# Cancer Genetics Risk Assessment and Counseling (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about cancer genetics risk assessment and counseling. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Executive Summary

This executive summary reviews the topics covered in this PDQ summary on cancer genetics risk assessment and genetic counseling, with hyperlinks to detailed sections below that describe the evidence on each topic.

- Identification of Individuals for Cancer Genetics Risk Assessment and Counseling
  Individuals are considered to be candidates for cancer risk assessment if they have a personal and/or family history (on the maternal or paternal side) or clinical characteristics with features suggestive of hereditary cancer. These features vary by type of cancer and specific hereditary syndrome. Criteria have been published to help identify individuals who may benefit from genetic counseling. It is important that individuals who are candidates for genetic testing undergo genetic education and counseling before testing to facilitate informed decision-making and adaptation to the risk or condition. Genetic education and counseling allow individuals to understand the risks, benefits, and limitations of genetic testing. This also allows individuals to consider possible medical uncertainties, cancer diagnoses, and/or medical management plans that accompany certain genetic test results.
- Components of Cancer Genetics Risk Assessment and Counseling
  Comprehensive cancer risk assessment and counseling is a consultative service that includes clinical assessment, genetic testing when appropriate, and risk management recommendations delivered in the context of one or more genetic counseling sessions. Pretest genetic counseling is an important part of the risk assessment process and helps patients understand their genetic testing options and potential outcomes. Posttest genetic counseling helps patients understand their test results, including the medical implications for themselves and their relatives.
  The recommended provision of cancer risk assessment services optimally involves care providers from multiple disciplines, including a genetic counselor; a genetics advanced practice nurse; a medical geneticist or a physician, such as an oncologist, surgeon, or internist; and potential referrals to other specialists, such as mental health professionals, endocrinologists, and reproductive specialists.
  Traditionally, genetic counseling services have been delivered using individualized, in-person appointments. However, other methodologies are being increasingly utilized, including group sessions, telephone counseling, and telemedicine by videoconferencing.
- Genetic Testing Considerations
  There are many factors that can influence an individual’s decision to undergo genetic testing and which type of test to use, including the presence of a known pathogenic variant in the family, patterns of cancer in the family, insurance coverage, family planning considerations, and the psychological impact of a test result. Previously, most germline genetic testing was offered for a single gene at a time; however, recent technological advances have resulted in the widespread availability of multigene (panel) testing, which can simultaneously test for pathogenic variants in many genes at once, often at costs comparable to single-gene testing. Research has examined the use and outcomes of multigene testing.
  Some health-related cancer genetic tests are also offered as direct-to-consumer (DTC) tests. While these tests may promote access and patient autonomy, the process may not include genetic counseling or interpretation of the results by a genetics professional. In addition, these tests may be incomplete or require confirmation with a second DNA sample sent to another clinical laboratory.
  Cascade genetic testing can be effective in identifying carriers of a pathogenic variant prior to cancer presentation which provides opportunities for cancer prevention, early detection, risk reduction, and ultimately improved health outcomes.
  Various cancer genetic service delivery approaches are being used to facilitate greater access to genetic counseling and testing. These approaches have been utilized to streamline the process by which high-risk or affected individuals are identified and referred to specialty genetic services for additional evaluation. These service delivery models vary in the processes by which patients receive genetic education, counseling, and testing.
- Ethical, Legal, and Social Implications
  Having an understanding of the ethical, legal, and social implications regarding cancer genetic testing may influence the clinician’s response to the complex questions and issues that may arise during the process of risk assessment and counseling. There are several ethical and legal considerations that factor into decisions about what responsibility, if any, providers have to directly inform at-risk relatives about hereditary cancer risks. This section addresses duty to warn, including legal frameworks and available guidance from professional societies. Consultation with an ethicist, ethics committee, legal counsel, privacy officer, and when applicable, an institutional review board, may be warranted in certain disclosure situations.
  Employment and insurance discrimination are common concerns for individuals considering genetic testing. The Genetic Information Nondiscrimination Act of 2008 (GINA), a Federal law passed in 2008, protects against health insurance and employment discrimination on the basis of genetics information for most people; however, it does not apply to members of the military or to long-term care, disability, and life insurance provisions.

## Introduction

This summary describes current approaches of assessing and counseling people about their chances of having an inherited susceptibility to cancer. Genetic counseling is defined by the National Society of Genetic Counselors (https://www.nsgc.org/page/faqs#counseling) (NSGC) as helping people understand and adapt to the medical, psychological, and familial implications of genetic contributions to disease. Practice resources from NSGC are available to help providers determine hereditary cancer risk and understand guidelines for clinical management of this risk.[1,2]

Individuals are candidates for cancer risk assessment if they have personal and/or family histories (in maternal or paternal lineages) with features suggestive of hereditary cancer. These features vary by type of cancer and specific hereditary syndrome. Practice resources have been published to help clinicians identify individuals who may benefit from a genetics evaluation and/or genetic counseling. Organizations like the National Comprehensive Cancer Network frequently update related genetic counseling and genetic testing guidelines.[3-6] The PDQ cancer genetics information summaries on breast, ovarian, endometrial, colorectal, prostate, kidney, and skin cancers and endocrine and neuroendocrine neoplasias describe the clinical features of hereditary syndromes associated with these conditions.

The following are features that suggest hereditary cancer:[7-11]

- Unusually early age of cancer onset (e.g., premenopausal breast cancer).
- Multiple primary cancers in a single individual (e.g., colorectal and endometrial cancer).
- Bilateral cancer in paired organs or multifocal disease (e.g., bilateral breast cancer or multifocal renal cancer).
- Clustering of the same type of cancer in close relatives (e.g., mother, daughter, and sisters with breast cancer).
- Cancers occurring in multiple generations of a family (i.e., autosomal dominant inheritance).
- Occurrence of rare tumors (e.g., retinoblastoma, adrenocortical carcinoma, granulosa cell tumor of the ovary, ocular melanoma, or duodenal cancer).
- Occurrence of epithelial ovarian, fallopian tube, or primary peritoneal cancer.
- Unusual presentation of cancer (e.g., male breast cancer).
- Uncommon tumor histology (e.g., medullary thyroid carcinoma).
- Rare cancers associated with birth defects (e.g., Wilms tumor and genitourinary abnormalities).
- Geographic or ethnic populations known to be at high risk of hereditary cancers. Genetic testing candidates may be identified based solely on ethnicity when a strong founder effect is present in a given population (e.g., Ashkenazi heritage and BRCA1/BRCA2 pathogenic variants).

As part of the process of genetic education and counseling, genetic testing may be considered when the following factors are present:[12-14]

- An individual's personal history (including ethnicity) and/or family history are suspicious for a genetic predisposition to cancer.
- The genetic test has sufficient sensitivity and specificity to be interpreted.
- The test will impact the individual's diagnosis, cancer management or cancer risk management, and/or help clarify risk in family members.

It is important that genetic testing candidates undergo genetic education and counseling prior to testing. This process allows greater understanding of disease risk and helps facilitate informed decision making.[3,4,10-14] Genetic education and counseling allow individuals to understand the risks, benefits, and limitations of genetic testing. This also allows individuals to consider possible medical uncertainties, cancer diagnoses, and/or medical management plans that accompany certain genetic test results.

### References

Berliner JL, Cummings SA, Boldt Burnett B, et al.: Risk assessment and genetic counseling for hereditary breast and ovarian cancer syndromes-Practice resource of the National Society of Genetic Counselors. J Genet Couns 30 (2): 342-360, 2021.33410258
Holter S, Hall MJ, Hampel H, et al.: Risk assessment and genetic counseling for Lynch syndrome - Practice resource of the National Society of Genetic Counselors and the Collaborative Group of the Americas on Inherited Gastrointestinal Cancer. J Genet Couns 31 (3): 568-583, 2022.35001450
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 2.2024. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed September 18, 2024.
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Colorectal. Version 1.2023. Plymouth Meeting, PA: National Comprehensive Cancer Network, 2023. Available with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_colon.pdf) Last accessed June 28, 2023.
Hampel H, Bennett RL, Buchanan A, et al.: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 17 (1): 70-87, 2015.25394175
Bashford MT, Kohlman W, Everett J, et al.: Addendum: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 21 (12): 2844, 2019.31332281
Tobias DH, Eng C, McCurdy LD, et al.: Founder BRCA 1 and 2 mutations among a consecutive series of Ashkenazi Jewish ovarian cancer patients. Gynecol Oncol 78 (2): 148-51, 2000.10926794
Beller U, Halle D, Catane R, et al.: High frequency of BRCA1 and BRCA2 germline mutations in Ashkenazi Jewish ovarian cancer patients, regardless of family history. Gynecol Oncol 67 (2): 123-6, 1997.9367693 98035842
Gabai-Kapara E, Lahad A, Kaufman B, et al.: Population-based screening for breast and ovarian cancer risk due to BRCA1 and BRCA2. Proc Natl Acad Sci U S A 111 (39): 14205-10, 2014.25192939
Randall LM, Pothuri B, Swisher EM, et al.: Multi-disciplinary summit on genetics services for women with gynecologic cancers: A Society of Gynecologic Oncology White Paper. Gynecol Oncol 146 (2): 217-224, 2017.28596016
Committee on Practice Bulletins–Gynecology, Committee on Genetics, Society of Gynecologic Oncology: Practice Bulletin No 182: Hereditary Breast and Ovarian Cancer Syndrome. Obstet Gynecol 130 (3): e110-e126, 2017.28832484
Robson ME, Storm CD, Weitzel J, et al.: American Society of Clinical Oncology policy statement update: genetic and genomic testing for cancer susceptibility. J Clin Oncol 28 (5): 893-901, 2010.20065170
Lancaster JM, Powell CB, Chen LM, et al.: Society of Gynecologic Oncology statement on risk assessment for inherited gynecologic cancer predispositions. Gynecol Oncol 136 (1): 3-7, 2015.25238946
Robson ME, Bradbury AR, Arun B, et al.: American Society of Clinical Oncology Policy Statement Update: Genetic and Genomic Testing for Cancer Susceptibility. J Clin Oncol 33 (31): 3660-7, 2015.26324357

## Identification of Candidates for Referral to Genetic Counseling

After an individual’s personal and family cancer histories have been collected, several factors could warrant referral to a genetics professional for evaluation of hereditary cancer syndromes. The American College of Medical Genetics and Genomics (ACMG) and the National Society of Genetic Counselors (NSGC) have published a comprehensive set of personal and family history criteria (https://www.nature.com/articles/gim2014147#recommendations) to guide the identification of at-risk individuals and appropriate referral for cancer genetic risk consultation.[1] These practice guidelines address tumor types, other potential features, and related criteria that would prompt a genetics referral. ACMG and NSGC state that the guidelines are intended to maximize appropriate referral of at-risk individuals for cancer genetics consultations, but they are not meant to provide genetic testing or treatment recommendations. Furthermore, ACMG and NSGC acknowledge other sources that provide updated and evolving genetic testing criteria (e.g., the National Comprehensive Cancer Network [NCCN]) and the increasing role of nongenetics professionals in facilitating genetic testing, especially to guide cancer treatment.[2] For more information, see the Cancer Genetics Service Delivery section.

### Tools to Identify Candidates for Genetic Counseling and Genetic Testing

All major societies recommend genetic services for patients at a moderate or high risk of having a hereditary cancer syndrome. In addition to published guidelines available through professional organizations,[2-5] there are also red flag cards, paper-based checklists, chatbots, and patient-directed online referral tools to identify patients who are candidates for genetic counseling and genetic testing. There are a number of commercially available tools (not addressed in this summary) that also offer risk assessment and/or facilitate genetic evaluation. These brief and simple screening tools may be administered to patients in a provider's waiting room or online prior to a visit. Some tools are publicly available and can be accessed directly by patients. For a list of some of these tools, see the table on Risk Assessment Information and the table on Online Pathogenic Variant Prediction Programs in Cancer Genetics Overview.

Many of these tools assess common features suggestive of hereditary cancer, but there are limitations. For example, there is variability in the tools' abilities to flag at-risk individuals based on extensive criteria, as outlined by current professional society guidelines (e.g., NCCN). Hence, some people who are candidates for genetic counseling and genetic testing will be missed by these tools. This includes individuals who may be considered low-risk based on these screening tools. Because of the potential clinical utility of genetic testing, clinical judgement may still be needed to determine the appropriateness of genetic counseling and testing in these individuals. Thus, clinical review of information on screening forms is still warranted.

Additional tools are available to assess the risk of harboring a specific pathogenic variant in a cancer susceptibility gene. For more information, see the Models for Prediction of Breast and Gynecologic Cancer Risk section in Genetics of Breast and Gynecologic Cancers and the Clinical risk assessment models that predict the likelihood of an MMR gene pathogenic variant section in Genetics of Colorectal Cancer.

### References

Hampel H, Bennett RL, Buchanan A, et al.: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 17 (1): 70-87, 2015.25394175
Bashford MT, Kohlman W, Everett J, et al.: Addendum: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 21 (12): 2844, 2019.31332281
Lancaster JM, Powell CB, Chen LM, et al.: Society of Gynecologic Oncology statement on risk assessment for inherited gynecologic cancer predispositions. Gynecol Oncol 136 (1): 3-7, 2015.25238946
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 2.2024. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed September 18, 2024.
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Colorectal. Version 1.2023. Plymouth Meeting, PA: National Comprehensive Cancer Network, 2023. Available with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_colon.pdf) Last accessed June 28, 2023.

## Cancer Risk Assessment and Counseling

Comprehensive cancer risk assessment is a consultative service that includes clinical assessment, genetic testing when appropriate, and risk management recommendations delivered in the context of one or more genetic counseling sessions. Pretest genetic counseling is an important part of the risk assessment process and helps patients understand their genetic testing options and potential outcomes. Posttest genetic counseling helps patients understand their test results, including the medical implications for themselves and their relatives.

The following professional organizations emphasize the importance of genetic counseling in the cancer risk assessment and genetic testing process:

- American College of Medical Genetics and Genomics.[1,2]
- American College of Obstetrics and Gynecology.[3]
- American Society of Clinical Oncology.[4]
- International Society of Nurses in Genetics.[5,6]
- National Society of Genetic Counselors.[7,8]
- National Comprehensive Cancer Network.[9,10]
- Oncology Nursing Society.[11]
- Society of Gynecologic Oncologists.[12,13]
- U.S. Preventive Services Task Force.[14]

For a list of organizations that have published clinical practices guidelines related to genetic counseling, risk assessment, genetic testing, and/or management for hereditary breast and gynecologic cancers, see the Indications for hereditary breast and gynecologic cancers genetic testing section in Genetics of Breast and Gynecologic Cancers.

Genetic counseling informs the consultand about potential cancer risks and the benefits and limitations of genetic testing and offers an opportunity to consider the potential medical, psychological, familial, and social implications of genetic information.[7,15] Descriptions of genetic counseling and the specialized practice of cancer risk assessment counseling are detailed below.

### Genetic Counseling

Genetic counseling has been defined by the National Society of Genetic Counselors as the process of helping people understand and adapt to the medical, psychological, and familial implications of genetic contributions to disease, including the following:[7]

- How inherited diseases and conditions might affect them or their families.
- How family and medical histories may impact the chance of disease occurrence or recurrence.
- Which genetic tests may or may not be right for them, and what those tests may or may not tell.
- How to make the most informed choices about health care conditions and risk.

Central to the philosophy and practice of genetic counseling are the principles of voluntary utilization of services, informed decision making, attention to psychosocial and affective dimensions of coping with genetic risk, and protection of patient confidentiality and privacy. This is facilitated through a combination of rapport building and information gathering; establishing or verifying diagnoses; risk assessment and calculation of quantitative occurrence/recurrence risks; education and informed consent processes; psychosocial assessment, support, and counseling appropriate to a family’s culture and ethnicity; and other relevant background characteristics.[16] The psychosocial assessment is especially important in the genetic counseling process because individuals most vulnerable to adverse effects of genetic information may include those who have had difficulty dealing with stressful life events in the past.[17] Variables that may influence psychosocial adjustment to genetic information include individual and familial factors; cultural factors; and health system factors such as the type of test, disease status, and risk information. Findings from a psychosocial assessment can be used to help guide the direction of the counseling session.[18] An important objective of genetic counseling is to provide an opportunity for shared decision making when the medical benefits of one course of action are not demonstrated to be superior to another. The relationship between the availability of effective medical treatment for carriers of pathogenic variants and the clinical validity of a given test affects the degree to which personal choice or physician recommendation is supported in counseling at-risk individuals.[19] Uptake of genetic counseling services among those referred varies based on the cancer syndrome and the clinical setting. Efforts to decrease barriers to service utilization are ongoing (e.g., the use of a patient navigator or an oncology clinic–based genetic counselor may increase utilization of these services).[20-22] Readers interested in the nature and history of genetic counseling are referred to a number of comprehensive reviews.[23-28]

### Pretest Genetic Education and Counseling Outcomes

Cancer risk assessment counseling has emerged as a specialized practice that requires knowledge of genetics, oncology, and individual and family counseling skills that may be provided by health care providers with this interdisciplinary training.[29] Some centers providing cancer risk assessment services involve a multidisciplinary team, which may include a genetic counselor; a genetics advanced practice nurse; a medical geneticist or a physician, such as an oncologist, surgeon, or internist; and a mental health professional.

### References

Hampel H, Bennett RL, Buchanan A, et al.: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 17 (1): 70-87, 2015.25394175
Bashford MT, Kohlman W, Everett J, et al.: Addendum: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 21 (12): 2844, 2019.31332281
Committee on Practice Bulletins–Gynecology, Committee on Genetics, Society of Gynecologic Oncology: Practice Bulletin No 182: Hereditary Breast and Ovarian Cancer Syndrome. Obstet Gynecol 130 (3): e110-e126, 2017.28832484
Robson ME, Bradbury AR, Arun B, et al.: American Society of Clinical Oncology Policy Statement Update: Genetic and Genomic Testing for Cancer Susceptibility. J Clin Oncol 33 (31): 3660-7, 2015.26324357
International Society of Nurses in Genetics: Provision of Quality Genetic Services and Care: Building a Multidisciplinary, Collaborative Approach among Genetic Nurses and Genetic Counselors. Pittsburgh, Pa: International Society of Nurses in Genetics, 2006. Available online (https://www.isong.org/resources/Documents/PS_Quality_Genetic_Services_Care.pdf). Last accessed December 9, 2024.
International Society of Nurses in Genetics: Genetic Counseling for Vulnerable Populations: The Role of Nursing. Pittsburgh, Pa: International Society of Nurses in Genetics, 2010. Available online (https://www.isong.org/resources/Documents/PS_Genetic_Counseling.pdf). Last accessed December 9, 2024.
Resta R, Biesecker BB, Bennett RL, et al.: A new definition of Genetic Counseling: National Society of Genetic Counselors' Task Force report. J Genet Couns 15 (2): 77-83, 2006.16761103
Berliner JL, Cummings SA, Boldt Burnett B, et al.: Risk assessment and genetic counseling for hereditary breast and ovarian cancer syndromes-Practice resource of the National Society of Genetic Counselors. J Genet Couns 30 (2): 342-360, 2021.33410258
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 2.2024. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed September 18, 2024.
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Colorectal. Version 1.2023. Plymouth Meeting, PA: National Comprehensive Cancer Network, 2023. Available with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_colon.pdf) Last accessed June 28, 2023.
Oncology nursing: the application of cancer genetics and genomics throughout the oncology care continuum. Oncol Nurs Forum 40 (1): 10-1, 2013.23269761
Lancaster JM, Powell CB, Chen LM, et al.: Society of Gynecologic Oncology statement on risk assessment for inherited gynecologic cancer predispositions. Gynecol Oncol 136 (1): 3-7, 2015.25238946
Randall LM, Pothuri B, Swisher EM, et al.: Multi-disciplinary summit on genetics services for women with gynecologic cancers: A Society of Gynecologic Oncology White Paper. Gynecol Oncol 146 (2): 217-224, 2017.28596016
Owens DK, Davidson KW, Krist AH, et al.: Risk Assessment, Genetic Counseling, and Genetic Testing for BRCA-Related Cancer: US Preventive Services Task Force Recommendation Statement. JAMA 322 (7): 652-665, 2019.31429903
Resta RG: Defining and redefining the scope and goals of genetic counseling. Am J Med Genet C Semin Med Genet 142C (4): 269-75, 2006.16878300
Accreditation Council for Genetic Counseling: Practice-Based Competencies for Genetic Counselors. Accreditation Council for Genetic Counseling, 2023. Available online (https://www.gceducation.org/wp-content/uploads/2024/08/ACGC_PracticeBasedCompetencies_2023.pdf). Last accessed December 9, 2024.
Hirschberg AM, Chan-Smutko G, Pirl WF: Psychiatric implications of cancer genetic testing. Cancer 121 (3): 341-60, 2015.25234846
Riley BD, Culver JO, Skrzynia C, et al.: Essential elements of genetic cancer risk assessment, counseling, and testing: updated recommendations of the National Society of Genetic Counselors. J Genet Couns 21 (2): 151-61, 2012.22134580
Burke W, Pinsky LE, Press NA: Categorizing genetic tests to identify their ethical, legal, and social implications. Am J Med Genet 106 (3): 233-40, 2001 Fall.11778984 21637257
Rahm AK, Sukhanova A, Ellis J, et al.: Increasing utilization of cancer genetic counseling services using a patient navigator model. J Genet Couns 16 (2): 171-7, 2007.17277995
Kentwell M, Dow E, Antill Y, et al.: Mainstreaming cancer genetics: A model integrating germline BRCA testing into routine ovarian cancer clinics. Gynecol Oncol 145 (1): 130-136, 2017.28162234
Kishan AU, Gomez CL, Dawson NA, et al.: Increasing Appropriate BRCA1/2 Mutation Testing: The Role of Family History Documentation and Genetic Counseling in a Multidisciplinary Clinic. Ann Surg Oncol 23 (Suppl 5): 634-641, 2016.27619940
Walker AP: The practice of genetic counseling. In: Baker DL, Schuette JL, Uhlmann WR, eds.: A Guide to Genetic Counseling. Wiley-Liss, 1998, pp 1-26.
Bartels DM, LeRoy BS, Caplan AL, eds.: Prescribing Our Future: Ethical Challenges in Genetic Counseling. Aldine De Gruyter, 1993.
Kenen RH: Genetic counseling: the development of a new interdisciplinary occupational field. Soc Sci Med 18 (7): 541-9, 1984.6719149 84196534
Kenen RH, Smith AC: Genetic counseling for the next 25 years: models for the future. J Genet Couns 4 (2): 115-24, 1995.
Biesecker BB: Goals of genetic counseling. Clin Genet 60 (5): 323-30, 2001.11903329 21913028
Weil Jon: Psychosocial Genetic Counseling. Oxford University Press, 2000.
Freedman AN, Wideroff L, Olson L, et al.: US physicians' attitudes toward genetic testing for cancer susceptibility. Am J Med Genet A 120A (1): 63-71, 2003.12794694

## Components of the Risk Assessment Process

This section provides an overview of critical elements in the cancer risk assessment process.

A number of professional guidelines on the elements of cancer genetics risk assessment and counseling are available.[1-5] Except where noted, the discussion below is based on these guidelines.

The cancer risk assessment and genetic counseling process consists of one or more consultative sessions and generally includes the following:

- A detailed, multifaceted assessment including medical, psychosocial, and family history.
- A determination of the risk of cancer and/or indication for genetic testing based on evidence of an inherited cancer syndrome.
- Education and counseling about familial/hereditary cancer risks.
- If appropriate, review of genetic testing options as well as potential limitations, risks, and benefits of testing.
- Establishment of a cancer risk management plan.
- Discussion of follow-up plans, provision of referrals, educational materials, etc.

### Assessment

At the outset of the initial counseling session, eliciting and addressing the consultand's perceptions and concerns about cancer and his or her expectations of the risk assessment process helps to engage the consultand in the session. This also helps inform the provider about practical or psychosocial issues and guides the focus of counseling and strategies for risk assessment.

#### Psychosocial assessment

The genetic counseling process that takes place as part of a cancer risk assessment can identify factors that contribute to the consultand's perception of cancer risk and motivations to seek cancer risk assessment and genetic testing. It can also identify potential psychological issues that may need to be addressed during or after the session, particularly after genetic testing. Information collected before and/or during the session may include the following:

- Motivations for seeking cancer risk assessment.
- Beliefs about the causes of cancer.
- Experiences with cancer and feelings, perceptions, concerns, or fears related to those experiences.
- The influence of cancer experiences and perceptions on health behaviors and cancer screening practices.
- Cultural, religious, and socioeconomic backgrounds.
- General psychological history, such as a history of depression/anxiety, medication use, and ongoing treatments for psychiatric illnesses.
- Coping mechanisms.
- Support systems.
- Cognitive deficits in the consultand, which may limit his/her understanding of the genetic information provided and/or hinder his/her ability to give informed consent.
- Patterns of communication within the family, including cohesion/closeness of family members (or lack thereof), and the family beliefs/values that affect health behaviors. Ethnic and cultural factors may also play an important role in guiding behavior in some families.
- The health of family members (i.e., new diagnoses of cancer or deaths from cancer) and their relationship statuses (i.e., divorced, married, grieving) may inform the provider about the timing of the individual’s participation in genetic counseling or testing. These factors may also reveal possible contraindications for genetic testing at the time of the patient’s genetic counseling session.

Either alone or in consultation with a mental health provider, health care providers offering cancer risk counseling attempt to assess whether there are factors suggesting risk of adverse psychological outcomes after disclosure of risk and/or genetic status.

#### Risk perception

Perceived risk can play an important role in an individual’s decision to participate in counseling,[6] despite the fact that perceived risk often varies substantially from statistical risk estimates.[7-9]

### Clinical Evaluation

#### Personal health history

Consideration of the consultand's personal health history is essential in cancer risk assessment, regardless of whether the individual has a personal history of cancer. Important information to obtain about the consultand's health history includes the following:[2,3]

- Current age.
- Race, ancestry, and ethnicity.
- History of benign or precancerous tumors or polyps, surgeries, biopsies, major illnesses, medications, and reproductive history (for women, this includes age at menarche, parity, age at first live birth, age at menopause, and history of exogenous hormone use).
- Screening practices and date of last screening exams, including imaging and/or physical examinations.
- Environmental exposures.
- Past and current alcohol intake and tobacco use.
- Diet, exercise, and complementary and alternative medicine practices may also be assessed.

For consultands with a history of cancer, additional information collected includes the following:

- Site/type of primary malignancy and any metastasis or recurrence.
- Age at diagnosis.
- Pathology findings/staging.
- Prior germline genetic testing results.
- Prior tumor testing results (including genomic profiling).[10,11] For more information on the implications of tumor testing, see the Clinical Sequencing section in Cancer Genetics Overview.
- Treatment (e.g., surgery, chemotherapy, radiation therapy, targeted therapy), including whether genetic risk assessment may affect treatment.
- Bilaterality of disease, if applicable.
- Current surveillance plan.
- Carcinogenic exposures (e.g., alcohol and tobacco use, sun exposure, radiation exposure, asbestos exposure) or other known cancer site-specific risk factors.
- How the cancer was detected (e.g., self-exam, screening test, presenting symptoms) may also be assessed.

#### Physical examination

In some cases, a physical exam is conducted by a qualified medical professional to determine whether the individual has physical findings suggestive of a hereditary cancer predisposition syndrome or to rule out evidence of an existing malignancy. For example, a medical professional may look for the sebaceous adenomas seen in Muir-Torre syndrome, measure the head circumference or perform a skin exam to rule out benign cutaneous features associated with Cowden syndrome, or perform a clinical breast and axillary lymph node exam on a woman undergoing a breast cancer risk assessment.

#### Family history

##### Documenting the family history

The family history is an essential tool for cancer risk assessment. Family history may be collected before or during a clinical encounter via an interview with a clinician. Self-administered family history collection tools are an alternative and may improve efficiency. A meta-analysis of 28 studies investigating 27 electronic family history tools reported that patients found these tools acceptable and efficient (average completion time, 31 minutes). This meta-analysis also showed that these tools had high completion rates (average completion rate, 86%) and were more comprehensive when compared with paper-based surveys and clinician interviews.[12] In these studies, family history collection occurred in one of two ways: 1) online before visits, or 2) in clinic via kiosks or electronic tablets. However, it was challenging to integrate tool-collected information into electronic medical records, and functionality was also an issue. Collecting family history from multiple relatives in a single family has been shown to increase the number of family members reported to have cancer, compared with family history information provided by a single family member.[13]

Details of the family health history are best summarized in the form of a family tree, or pedigree. The pedigree, a standardized graphic representation of family relationships, facilitates identification of patterns of disease transmission, recognition of the clinical characteristics associated with specific hereditary cancer syndromes, and determination of the best strategies and tools for risk assessment.[14,15]

Current standards of pedigree nomenclature have been published by the National Society of Genetic Counselors (NSGC) and adopted by the National Comprehensive Cancer Network. See these referenced works for detailed explanations, discussion, and examples of pedigree symbols.[10,16]

Documentation of a comprehensive family cancer history typically includes the following:

- A three-generation pedigree consisting of a minimum of first- and second-degree relatives on both the maternal and paternal sides of the family. Information on multiple generations helps to demonstrate inheritance patterns. Hereditary cancer can be inherited from either the maternal or the paternal side of the family, even in sex-limited (e.g., prostate cancer) and sex-influenced (e.g., breast cancer) phenotypes.[17]
- Race, ancestry, and ethnicity of all grandparents. This may influence decisions about genetic testing because specific pathogenic variants in some genes are known to occur with increased frequency in some populations (founder effect).[17]
- Information about seemingly unrelated conditions, such as birth defects, atypical skin bumps, or other nonmalignant conditions of children and adults that may aid in the diagnosis of a cancer susceptibility syndrome.
- Notation of adoption, nonpaternity (the biologic father should be included in the pedigree), consanguinity, and use of assisted reproductive technology (e.g., donor egg or sperm).
- Distinguish gender from sex in the pedigree when they are discordant.[16]

A three-generation family history includes the following:

- First-degree relatives (e.g., children, brothers and sisters, and parents).
- Second-degree relatives (e.g., grandparents, aunts and uncles, nieces and nephews, grandchildren, and half-siblings).
- Third-degree relatives (e.g., first cousins, great aunts, and great uncles).
- Additional distant relatives are included if information is available, especially when there are known cancer histories among them.

For any relative with cancer, collect the following information:[18]

- Primary site of each cancer. Obtaining medical documentation of key cancers (e.g., pathology reports, clinical documents, and death certificates) is especially relevant to risk assessment and/or management recommendations.
- Age at diagnosis for each primary cancer.
- Where the relative was diagnosed and/or treated.
- History of surgery or treatments that may have reduced the risk of cancer. For example, bilateral salpingo-oophorectomy in a premenopausal woman significantly reduces the risk of ovarian and breast cancers. This may mask underlying hereditary predisposition to these cancers.
- Current age (if living).
- Age at death and cause of death (if deceased).
- Carcinogenic exposures (e.g., alcohol and tobacco use, sun exposure, radiation exposure, asbestos exposure) or other known cancer site-specific risk factors.
- Prior germline genetic testing results.
- Other significant health problems.
- For more information, see the Accuracy of the family history section.

For relatives not affected with cancer, collect the following information:

- Current age or age at death.
- Cause of death (if deceased).
- History of any surgeries or treatments that may have reduced the risk of cancer.
- Cancer screening practices.
- Any nonmalignant features associated with the syndrome in question.
- Carcinogenic exposures (e.g., alcohol and tobacco use, sun exposure, radiation exposure, asbestos exposure) or other known cancer site-specific risk factors.
- Prior germline genetic testing results.
- Prior tumor testing results (including genomic profiling).
- Other significant health problems.

##### Accuracy of the family history

The accuracy of the family history has a direct bearing on determining the differential diagnoses, selecting appropriate testing, interpreting results of the genetic tests, refining individual cancer risk estimates, and outlining screening and risk reduction recommendations. People often have incomplete or inaccurate information about the cancer history in their families.[15,18-25] In a nationally representative sample of 3,504 adults from the United States, only 31% of participants stated that they knew the cancers in their relatives very well.[26] Accuracy of family history reporting varied by cancer site and a relative's degree of relatedness to the patient.[23,27,28] Reporting of cancer family histories was the most accurate for breast cancer cases [23,28,29] and less accurate for gynecologic [23,28] and colon cancer cases.[23]

Self-reported family histories may contain errors, and in rare instances, they can be fictitious.[21,28,30] Obtaining a pathology report is the most reliable way to document a cancer's histology. Verification of cancers in a family history can also be achieved via other medical records, tumor registries, and/or death certificates. Patient education has been shown to improve the completeness of family history collection and may lead to more-accurate risk stratification, referrals for genetic counseling, and changes to management recommendations.[31] Confirming the primary site of cancers in the family that will affect the calculation of hereditary predisposition probabilities and/or estimation of empiric cancer risks may be important, especially if decisions about treatments such as risk-reducing surgery will be based on this family history.[21,30]

### Determining Cancer Risk

#### Analysis of the family history

Because a family history of cancer is one of the important predictors of cancer risk, analysis of the pedigree constitutes an important aspect of risk assessment. This analysis might be thought of as a series of the following questions:

- What evidence suggests that a cancer susceptibility syndrome is present in this family?
- If a syndrome is suspected, what are the differential diagnoses?
- What factors can make the family history difficult to interpret?
- What is the most likely mode of inheritance for a hereditary cancer syndrome?
- What is a family member's risk of developing cancer if an inherited susceptibility exists?
- If a recognizable hereditary cancer syndrome is not found, what is an individual's cancer risk based on other epidemiological risk factors?

1. What evidence suggests that a cancer susceptibility syndrome is present in this family?
  Hereditary cancer syndromes are found by analyzing both pedigrees and physical findings. The index of suspicion is raised by the following:[17]
  - Multiple cancers in close relatives, particularly in multiple generations.
  - Early age of cancer onset (younger than age 40 to 50 y for adult-onset cancers).
  - Multiple primary cancers in a single individual.
  - Bilateral cancers.
  - Recognition of the known association between etiologically related cancers in the family (e.g., breast and ovarian cancers; colon and endometrial cancers).
  - Presence of congenital anomalies or precursor lesions that are known to be associated with increased cancer risk (e.g., presence of atypical nevi and risk of malignant melanoma).
  - Recognizable mendelian inheritance pattern.
  - Specific tumor types or pathologies associated with germline pathogenic variants in cancer susceptibility genes, regardless of family history (e.g., ovarian cancer, medullary thyroid cancer, triple-negative breast cancer, sex cord tumors in ovarian cancer). For more information on these tumor types, see Genetics of Breast and Gynecologic Cancers and Genetics of Endocrine and Neuroendocrine Neoplasias.
  - Abnormal results from colon or endometrial tumor testing with microsatellite instability or immunohistochemistry, suggestive of Lynch syndrome. For more information, see the Genetics of Lynch syndrome section in Genetics of Colorectal Cancer.
  - Somatic variants identified from tumor genomic profiling that may be present in the germline.
  Clinical characteristics associated with different cancer genetic syndromes are summarized in the following comprehensive set of personal and family history criteria (https://www.nature.com/articles/gim2014147#recommendations) published by the American College of Medical Genetics and Genomics (ACMG) and the National Society of Genetic Counselors (NSGC).[32] These practice guidelines address tumor types, other potential features, and related criteria that would prompt a genetics referral. ACMG and NSGC state that the guidelines are intended to maximize appropriate referral of at-risk individuals for cancer genetics consultations, but they are not meant to provide genetic testing or treatment recommendations. However, these organizations also note the importance of consulting other guidelines that are more frequently updated, like the National Comprehensive Cancer Network.[33]
2. If a syndrome is suspected, what are the differential diagnoses?
  The most common indications for genetic counseling/testing are suspected hereditary breast cancer or hereditary colon cancer syndromes.
  For hereditary breast cancer, genetic counseling and testing criteria are broad.[10,32] Multigene panel testing has revealed that pathogenic variants in several other high- and moderate-penetrance genes other than BRCA1 and BRCA2 contribute to this phenotype, such as PALB2, CHEK2, and ATM.
  Differential diagnoses for hereditary colon cancer syndromes are based on several factors, including the following: number of colorectal polyps, type of colorectal polyps, histopathology of gastrointestinal malignancies, and histopathology of other malignancies.[34,35] However, in the absence of polyposis and rare pathologies, Lynch syndrome is often on the differential diagnosis list. Furthermore, Lynch syndrome may be on the differential diagnosis list when there are cases of breast and/or ovarian cancer in the family that are not consistent with hereditary breast and ovarian cancer.[36,37] For more information, see the Lynch syndrome section in Genetics of Colorectal Cancer.
  Diagnostic and testing criteria exist for several rare syndromes such as Li-Fraumeni syndrome,[38] Cowden syndrome,[39,40] multiple endocrine neoplasias,[41] and familial adenomatous polyposis.[10,34] In some cases, pathognomonic features are indicators for rare cancer syndromes.[39,40]
  Based on these considerations, genetic testing options include targeted testing for pathogenic variants in one or several genes or testing with a large gene panel.
3. What factors can make the family history difficult to interpret?
  Other factors may complicate recognition of basic inheritance patterns or represent different types of disease etiology.[42-44]
  Common examples of factors that complicate family history structure include the following:
  - Small family size.
  - Incomplete information due to a lack of family history knowledge (e.g., due to adoption or lack of information about cancers in relatives).
  - Gender imbalance (e.g., few women in a family suspected of hereditary breast cancer).
  - Deaths at particularly early ages.
  - Removal of the at-risk organ, either for risk reduction or as a result of a medical condition (e.g., hysterectomy due to history of uterine fibroids or endometriosis may hamper the identification of Lynch syndrome).
  - Misattributed parentage.
  - Consanguinity.
  Genetic factors that may affect family history interpretation include:
  - Late or variable onset of disease.
  - Nonpenetrance.
  - Variable expression.
  - Genetic heterogeneity.
  - De novo pathogenic variant.
  - Mosaicism (somatic or germline).
4. What is the most likely mode of inheritance for a hereditary cancer syndrome?
  The mode of inheritance refers to the way that genetic traits are transmitted in a family.
  Most modes of inheritance are established when the patient is given a clinical diagnosis and when a compatible, but not necessarily conclusive, inheritance pattern is seen on a pedigree.[45] Most recognized hereditary cancer syndromes are inherited in an autosomal dominant or an autosomal recessive fashion. Clues to recognizing these patterns within a pedigree are described below.
  Autosomal dominant
  - Autosomal dominant inheritance refers to disorders that are expressed in heterozygotes (i.e., the affected person has one copy of a pathogenic variant and one normal copy of the gene). All of the major hereditary breast/gynecological and colorectal cancer syndromes are inherited in an autosomal dominant fashion; these syndromes include the following: BRCA1- and BRCA2-associated hereditary breast and gynecologic cancers, Li-Fraumeni syndrome, Cowden syndrome, Lynch syndrome. Autosomal dominant inheritance is characterized by the following factors:
    - Vertical occurrence (i.e., syndrome-associated cancers are seen in successive generations).
    - Syndrome-associated cancers are seen only on one side of the family (i.e., unipaternal or unimaternal).
    - Males and females may inherit and transmit the disorder to offspring.
    - Male-to-male transmission may be seen.
    - Offspring have a 50% chance of inheriting a pathogenic variant and a 50% chance of inheriting a normal copy of the gene.
    - The condition may appear to skip a generation due to several factors: incomplete penetrance, early death, delayed age of disease onset, or a small number of affected males/females when the at-risk organ is gender-specific (e.g., prostate and ovary).
    - It is possible for an individual to have a de novo (new) pathogenic variant. This person would be the first affected member of his or her family, but he/she could transmit this pathogenic variant to his/her offspring in an autosomal dominant fashion.
    - It is possible for an individual to have pathogenic variants in more than one gene associated with known autosomal dominant inherited cancer predisposition syndromes. In families with phenotypes suggestive of more than one type of hereditary cancer syndrome, identifying multiple pathogenic variants helps better explain complex personal and/or family histories of cancer. This can help determine the appropriate testing strategy for family members.[46]
  Autosomal recessive
  - In autosomal recessive inheritance, an affected person must be homozygous (i.e., an individual has two pathogenic variants and inherited one pathogenic variant from each parent). Well-defined cancer susceptibility syndromes with autosomal recessive inheritance patterns include the following: Bloom syndrome, ataxia telangiectasia, MUTYH-associated polyposis, and Fanconi anemia. Autosomal recessive inheritance is characterized by the following:
    - Horizontal occurrence (i.e., syndrome-associated cancers are only seen in one generation; affected siblings are seen in the absence of affected parents). This is generally not seen in successive generations.
    - Pathogenic variants are inherited from both sides of the family (i.e., biparental inheritance).
    - Parents are heterozygous carriers; each parent carries one pathogenic variant and one functional copy of the gene.
    - Parents usually do not express the features associated with the pathogenic variant that they carry; in some cases, parents may show a mild version of some features.
    - When two parents are heterozygous, there is a 25% risk for future offspring to be affected (homozygous).
  Complex inheritance
  - Most cancers, and most familial cancers, appear to have a complex etiology. Within clinical settings, negative or uninformative genetic testing results are common. Multiple factors may contribute to the development of the observed cancer(s); these factors may be difficult to pinpoint.
  - Complex or multifactorial disease inheritance is used to describe conditions caused by genetic and environmental factors. In contrast to mendelian diseases, where carrying one pathogenic variant is associated with a high likelihood for developing the disease, complex/multifactorial diseases are caused by the interaction of genes and environmental factors. Therefore, a single genetic locus is not responsible for the condition. In most cases, the combined effects of genetic, lifestyle, and environmental factors determine a person’s likelihood of being affected with a condition, such as cancer.
    Clustering of cancer among relatives is common. However, determining the underlying causes of this is difficult when there is not a clear pattern of cancer in the family. Individuals with common malignancies, like lung cancer, can have many relatives with cancer. These familial aggregations are thought to be caused by a combination of the following: exposures to known carcinogens (such as tobacco smoke), pathogenic variants in high-penetrance cancer risk genes, and alterations in low-penetrance genes that affect the metabolism of carcinogens.[47]
    The general practitioner is likely to encounter some families with strong genetic predispositions to cancer. Recognizing an individual's cancer susceptibility may have dramatic consequences for his/her health and management. Although some high-risk pathogenic variants in major cancer susceptibility genes are consistent with recognizable mendelian inheritance patterns, these syndromes are rare.
5. What is a family member's risk of developing cancer if an inherited susceptibility exists?
  These probabilities vary by syndrome, family, gene, and pathogenic variant. Different pathogenic variants in the same gene can confer varying cancer risks, or the same pathogenic variant can be associated with different clinical manifestations in separate families. Many of these scenarios can be attributed to penetrance and expressivity. For more information, see the Penetrance of Inherited Susceptibility to Hereditary Breast and/or Gynecologic Cancers section in Genetics of Breast and Gynecologic Cancers.
6. If a recognizable hereditary cancer syndrome is not found, what is an individual's cancer risk based on other epidemiological risk factors?
  A positive family history may provide information about cancer risk, even when a hereditary cancer syndrome is not found. For example, the risk of having a single relative affected with breast or colorectal cancer can be estimated from epidemiologic data and family studies. For more information, see Genetics of Breast and Gynecologic Cancers and Genetics of Colorectal Cancer.

#### Methods of quantifying cancer risk

The overarching goal of cancer risk assessment is to individualize cancer risk management recommendations based on personalized risk. Methods to calculate risk utilize health history information and risk factor and family history data often in combination with emerging biologic and genetic/genomic evidence to establish predictions.[48] Multiple methodologies are used to calculate risk, including statistical models, prevalence data from specific populations, penetrance data when a documented pathogenic variant has been identified in a family, mendelian inheritance, and Bayesian analysis. All models have distinct capabilities, weaknesses, and limitations based on the methodology, sample size, and/or population used to create the model. Methods to individually quantify risk encompass two primary areas: the probability of harboring a pathogenic variant in a cancer susceptibility gene and the risk of developing a specific form of cancer.[48]

##### Risk of harboring a pathogenic variant in a cancer susceptibility gene

The decision to offer genetic testing for cancer susceptibility is complex and can be aided in part by objectively assessing an individual's and/or family's probability of harboring a pathogenic variant.[49] Predicting the probability of harboring a pathogenic variant in a cancer susceptibility gene can be done using several strategies, including empiric data, statistical models, population prevalence data, Mendel’s laws, Bayesian analysis, and specific health information, such as tumor-specific features.[49,50] All of these methods are gene specific or cancer-syndrome specific and are employed only after a thorough assessment has been completed and genetic differential diagnoses have been established.

If a gene or hereditary cancer syndrome is suspected, syndrome-specific models can be used to determine if genetic testing is warranted. Models and prevalence data are most effective when they are applied to the populations that are best suited for their use. For instance, a model or prevalence data derived from a population study of individuals older than 35 years may not accurately be applied in a population aged 35 years and younger. Care must be taken when interpreting the data obtained from various risk models because they differ with regard to what is actually being estimated. Some models estimate the risk of a pathogenic variant being present in the family; others estimate the risk of a pathogenic variant being present in the individual being counseled. Some models estimate the risk of specific cancers developing in an individual, while others estimate more than one of the data above. Other important considerations include critical family constructs, which can significantly impact model reliability, such as small family size or male-dominated families when the cancer risks are predominantly female in origin, adoption, and early deaths from other causes.[42,50] In addition, most models provide gene and/or syndrome-specific probabilities but do not account for the possibility that the personal and/or family history of cancer may be conferred by an as-yet-unidentified cancer susceptibility gene.[43] In the absence of a documented pathogenic variant in the family, critical assessment of the personal and family history is essential in determining the usefulness and limitations of probability estimates used to aid in the decisions regarding indications for genetic testing.[43,49,50]

For more information on syndrome-specific models, see the following summaries:

- Genetics of Breast and Gynecologic Cancers
- Genetics of Colorectal Cancer
- Genetics of Skin Cancer

When a pathogenic variant has been identified in a family and a test report documents that finding, prior probabilities can be ascertained with a greater degree of reliability. In this setting, probabilities can be calculated based on the pattern of inheritance associated with the gene in which the pathogenic variant has been identified. In addition, critical to the application of mendelian inheritance is the consideration of integrating Bayes Theorem, which incorporates other variables, such as current age, into the calculation for a more accurate posterior probability.[51,52] This is especially useful in individuals who have lived to be older than the age at which cancer is likely to develop based on the pathogenic variant identified in their family and therefore have a lower likelihood of harboring the family pathogenic variant when compared with the probability based on their relationship to the carrier in the family.

Even in the case of a documented pathogenic variant on one side of the family, careful assessment and evaluation of the individual’s personal and family history of cancer is essential to rule out cancer risk or suspicion of a cancer susceptibility gene pathogenic variant on the other side of the family (maternal or paternal, as applicable).[53] Segregation of more than one pathogenic variant in a family is possible (e.g., in circumstances in which a cancer syndrome has founder pathogenic variants associated with families of particular ancestral origin).

##### Risk of developing cancer

Unlike pathogenic variant probability models that predict the likelihood that a given personal and/or family history of cancer could be associated with a pathogenic variant in a specific gene(s), other methods and models can be used to estimate the risk of developing cancer over time. Similar to pathogenic variant probability assessments, cancer risk calculations are also complex and necessitate a detailed health history and family history. In the presence of a documented pathogenic variant, cancer risk estimates can be derived from peer-reviewed penetrance data. Penetrance data are constantly being refined and many genetic variants have variable penetrance because other variables may impact the absolute risk of cancer in any given patient. Modifiers of cancer risk in carriers of pathogenic variants include the variant's effect on the function of the gene/protein (e.g., variant type and position), the contributions of modifier genes, and personal and environmental factors (e.g., the impact of bilateral salpingo-oophorectomy performed for other indications in a woman who harbors a BRCA pathogenic variant).[54] When there is evidence of an inherited susceptibility to cancer but genetic testing has not been performed, analysis of the pedigree can be used to estimate cancer risk. This type of calculation uses the probability the individual harbors a genetic variant and variant-specific penetrance data to calculate cancer risk.[51]

In the absence of evidence of a hereditary cancer syndrome, several methods can be utilized to estimate cancer risk. Relative risk data from studies of specific risk factors provide ratios of observed versus expected cancers associated with a given risk factor. However, utilizing relative risk data for individualized risk assessment can have significant limitations: relative risk calculations will differ based on the type of control group and other study-associated biases, and comparability across studies can vary widely.[52] In addition, relative risks are lifetime ratios and do not provide age-specific calculations, nor can the relative risk be multiplied by population risk to provide an individual's risk estimate.[52,55]

In spite of these limitations, disease-specific cumulative risk estimates are most often employed in clinical settings. These estimates usually provide risk for a given time interval and can be anchored to cumulative risks of other health conditions in a given population (e.g., the 5-year risk by the Gail model).[52,55] Cumulative risk models have limitations that may underestimate or overestimate risk. For example, the Gail model excludes paternal family histories of breast cancer.[50] Furthermore, many of these models were constructed from data derived from predominantly white populations and may have limited validity when used to estimate risk in other ethnicities.[56]

Cumulative risk estimates are best used when evidence of other underlying significant risk factors have been ruled out. Careful evaluation of an individual's personal health and family history can identify other confounding risk factors that may outweigh a risk estimate derived from a cumulative risk model. For example, a woman with a prior biopsy showing lobular carcinoma in situ (LCIS) whose mother was diagnosed with breast cancer at age 65 years has a greater lifetime risk from her history of LCIS than her cumulative lifetime risk of breast cancer based on one first-degree relative.[57,58] In this circumstance, recommendations for cancer risk management would be based on the risk associated with her LCIS. Unfortunately, there is no reliable method for combining all of an individual's relevant risk factors for an accurate absolute cancer risk estimate, nor are individual risk factors additive.

In summary, careful ascertainment and review of personal health and cancer family history are essential adjuncts to the use of prior probability models and cancer risk assessment models to assure that critical elements influencing risk calculations are considered.[49] Influencing factors include the following:

- Differential diagnosis that is consistent with the personal and cancer family history.
- Consideration of factors that influence how informative the family history may be.
- Population that is best suited for the use of the model.
- Tumor-specific features that may be suspicious for an inherited predisposition or modify individual cancer risk predictions.
- Model-specific limitations that can overestimate or underestimate calculations.[43]

A number of investigators are developing health care provider decision support tools such as the Genetic Risk Assessment on the Internet with Decision Support (GRAIDS),[59] but at this time, clinical judgment remains a key component of any prior probability or absolute cancer risk estimation.[49]

### References

Robson ME, Bradbury AR, Arun B, et al.: American Society of Clinical Oncology Policy Statement Update: Genetic and Genomic Testing for Cancer Susceptibility. J Clin Oncol 33 (31): 3660-7, 2015.26324357
Berliner JL, Cummings SA, Boldt Burnett B, et al.: Risk assessment and genetic counseling for hereditary breast and ovarian cancer syndromes-Practice resource of the National Society of Genetic Counselors. J Genet Couns 30 (2): 342-360, 2021.33410258
Holter S, Hall MJ, Hampel H, et al.: Risk assessment and genetic counseling for Lynch syndrome - Practice resource of the National Society of Genetic Counselors and the Collaborative Group of the Americas on Inherited Gastrointestinal Cancer. J Genet Couns 31 (3): 568-583, 2022.35001450
Lancaster JM, Powell CB, Chen LM, et al.: Society of Gynecologic Oncology statement on risk assessment for inherited gynecologic cancer predispositions. Gynecol Oncol 136 (1): 3-7, 2015.25238946
Committee on Practice Bulletins–Gynecology, Committee on Genetics, Society of Gynecologic Oncology: Practice Bulletin No 182: Hereditary Breast and Ovarian Cancer Syndrome. Obstet Gynecol 130 (3): e110-e126, 2017.28832484
Rimer BK, Schildkraut JM, Lerman C, et al.: Participation in a women's breast cancer risk counseling trial. Who participates? Who declines? High Risk Breast Cancer Consortium. Cancer 77 (11): 2348-55, 1996.8635106 96224904
Evans DG, Burnell LD, Hopwood P, et al.: Perception of risk in women with a family history of breast cancer. Br J Cancer 67 (3): 612-4, 1993.8439512 93176708
Kash KM, Holland JC, Halper MS, et al.: Psychological distress and surveillance behaviors of women with a family history of breast cancer. J Natl Cancer Inst 84 (1): 24-30, 1992.1738170 92148846
Davis S, Stewart S, Bloom J: Increasing the accuracy of perceived breast cancer risk: results from a randomized trial with Cancer Information Service callers. Prev Med 39 (1): 64-73, 2004.15207987
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 2.2024. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed September 18, 2024.
Kuzbari Z, Bandlamudi C, Loveday C, et al.: Germline-focused analysis of tumour-detected variants in 49,264 cancer patients: ESMO Precision Medicine Working Group recommendations. Ann Oncol 34 (3): 215-227, 2023.36529447
Li X, Kahn RM, Wing N, et al.: Leveraging Health Information Technology to Collect Family Cancer History: A Systematic Review and Meta-Analysis. JCO Clin Cancer Inform 5: 775-788, 2021.34328789
Tehranifar P, Wu HC, Shriver T, et al.: Validation of family cancer history data in high-risk families: the influence of cancer site, ethnicity, kinship degree, and multiple family reporters. Am J Epidemiol 181 (3): 204-12, 2015.25568166
Bennett RL, Steinhaus KA, Uhrich SB, et al.: Recommendations for standardized human pedigree nomenclature. Pedigree Standardization Task Force of the National Society of Genetic Counselors. Am J Hum Genet 56 (3): 745-52, 1995.7887430
Bennett RL, French KS, Resta RG, et al.: Standardized human pedigree nomenclature: update and assessment of the recommendations of the National Society of Genetic Counselors. J Genet Couns 17 (5): 424-33, 2008.18792771
Bennett RL, French KS, Resta RG, et al.: Practice resource-focused revision: Standardized pedigree nomenclature update centered on sex and gender inclusivity: A practice resource of the National Society of Genetic Counselors. J Genet Couns 31 (6): 1238-1248, 2022.36106433
Lu KH, Wood ME, Daniels M, et al.: American Society of Clinical Oncology Expert Statement: collection and use of a cancer family history for oncology providers. J Clin Oncol 32 (8): 833-40, 2014.24493721
Schneider K: Collection and interpretation of cancer histories. In: Schneider KA: Counseling About Cancer: Strategies for Genetic Counseling. 2nd ed. Wiley-Liss, 2002, pp 129-166.
Mitchell RJ, Brewster D, Campbell H, et al.: Accuracy of reporting of family history of colorectal cancer. Gut 53 (2): 291-5, 2004.14724166
Schneider KA, DiGianni LM, Patenaude AF, et al.: Accuracy of cancer family histories: comparison of two breast cancer syndromes. Genet Test 8 (3): 222-8, 2004.15727243
Douglas FS, O'Dair LC, Robinson M, et al.: The accuracy of diagnoses as reported in families with cancer: a retrospective study. J Med Genet 36 (4): 309-12, 1999.10227399
Sijmons RH, Boonstra AE, Reefhuis J, et al.: Accuracy of family history of cancer: clinical genetic implications. Eur J Hum Genet 8 (3): 181-6, 2000.10780783
Mai PL, Garceau AO, Graubard BI, et al.: Confirmation of family cancer history reported in a population-based survey. J Natl Cancer Inst 103 (10): 788-97, 2011.21562245
Ozanne EM, O'Connell A, Bouzan C, et al.: Bias in the reporting of family history: implications for clinical care. J Genet Couns 21 (4): 547-56, 2012.22237666
Brennan P, Claber O, Brennan T: Cancer family history triage: a key step in the decision to offer screening and genetic testing. Fam Cancer 12 (3): 497-502, 2013.23238844
Krakow M, Rising CJ, Trivedi N, et al.: Prevalence and Correlates of Family Cancer History Knowledge and Communication Among US Adults. Prev Chronic Dis 17: E146, 2020.33211995
Qureshi N, Wilson B, Santaguida P, et al.: Collection and Use of Cancer Family History in Primary Care. Evidence Report/Technology Assessment No. 159. Agency for Healthcare Research and Quality, 2007. AHRQ Pub No. 08-E001.
Murff HJ, Spigel DR, Syngal S: Does this patient have a family history of cancer? An evidence-based analysis of the accuracy of family cancer history. JAMA 292 (12): 1480-9, 2004.15383520
John EM, Canchola AJ, Sangaramoorthy M, et al.: Race/Ethnicity and Accuracy of Self-Reported Female First-Degree Family History of Breast and Other Cancers in the Northern California Breast Cancer Family Registry. Cancer Epidemiol Biomarkers Prev 28 (11): 1792-1801, 2019.31488412
Evans DG, Kerr B, Cade D, et al.: Fictitious breast cancer family history. Lancet 348 (9033): 1034, 1996.8855883
Beadles CA, Ryanne Wu R, Himmel T, et al.: Providing patient education: impact on quantity and quality of family health history collection. Fam Cancer 13 (2): 325-32, 2014.24515581
Hampel H, Bennett RL, Buchanan A, et al.: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 17 (1): 70-87, 2015.25394175
Bashford MT, Kohlman W, Everett J, et al.: Addendum: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 21 (12): 2844, 2019.31332281
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Colorectal. Version 1.2023. Plymouth Meeting, PA: National Comprehensive Cancer Network, 2023. Available with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_colon.pdf) Last accessed June 28, 2023.
Spoto CPE, Gullo I, Carneiro F, et al.: Hereditary gastrointestinal carcinomas and their precursors: An algorithm for genetic testing. Semin Diagn Pathol 35 (3): 170-183, 2018.29397239
Roberts ME, Jackson SA, Susswein LR, et al.: MSH6 and PMS2 germ-line pathogenic variants implicated in Lynch syndrome are associated with breast cancer. Genet Med 20 (10): 1167-1174, 2018.29345684
Espenschied CR, LaDuca H, Li S, et al.: Multigene Panel Testing Provides a New Perspective on Lynch Syndrome. J Clin Oncol 35 (22): 2568-2575, 2017.28514183
Bougeard G, Renaux-Petel M, Flaman JM, et al.: Revisiting Li-Fraumeni Syndrome From TP53 Mutation Carriers. J Clin Oncol 33 (21): 2345-52, 2015.26014290
Pilarski R, Eng C: Will the real Cowden syndrome please stand up (again)? Expanding mutational and clinical spectra of the PTEN hamartoma tumour syndrome. J Med Genet 41 (5): 323-6, 2004.15121767
Eng C: PTEN Hamartoma Tumor Syndrome (PHTS). In: Adam MP, Feldman J, Mirzaa GM, et al., eds.: GeneReviews. University of Washington, Seattle, 1993-2024, pp. Available online (https://www.ncbi.nlm.nih.gov/books/NBK1488/). Last accessed May 8, 2025.
Brandi ML, Gagel RF, Angeli A, et al.: Guidelines for diagnosis and therapy of MEN type 1 and type 2. J Clin Endocrinol Metab 86 (12): 5658-71, 2001.11739416 21601881
Weitzel JN, Lagos VI, Cullinane CA, et al.: Limited family structure and BRCA gene mutation status in single cases of breast cancer. JAMA 297 (23): 2587-95, 2007.17579227
Kauff ND, Offit K: Modeling genetic risk of breast cancer. JAMA 297 (23): 2637-9, 2007.17579233
Kramer JL, Velazquez IA, Chen BE, et al.: Prophylactic oophorectomy reduces breast cancer penetrance during prospective, long-term follow-up of BRCA1 mutation carriers. J Clin Oncol 23 (34): 8629-35, 2005.16314625
Harper PS: Practical Genetic Counselling. 3rd ed. Wright, 1988.
Whitworth J, Skytte AB, Sunde L, et al.: Multilocus Inherited Neoplasia Alleles Syndrome: A Case Series and Review. JAMA Oncol 2 (3): 373-9, 2016.26659639
Stratton MR: Exploring the genomes of cancer cells: progress and promise. Science 331 (6024): 1553-8, 2011.21436442
Freedman AN, Seminara D, Gail MH, et al.: Cancer risk prediction models: a workshop on development, evaluation, and application. J Natl Cancer Inst 97 (10): 715-23, 2005.15900041
Lindor NM, Lindor RA, Apicella C, et al.: Predicting BRCA1 and BRCA2 gene mutation carriers: comparison of LAMBDA, BRCAPRO, Myriad II, and modified Couch models. Fam Cancer 6 (4): 473-82, 2007.17636425
Domchek SM, Eisen A, Calzone K, et al.: Application of breast cancer risk prediction models in clinical practice. J Clin Oncol 21 (4): 593-601, 2003.12586794 22474348
Riley BD, Culver JO, Skrzynia C, et al.: Essential elements of genetic cancer risk assessment, counseling, and testing: updated recommendations of the National Society of Genetic Counselors. J Genet Couns 21 (2): 151-61, 2012.22134580
Offit K, Brown K: Quantitating familial cancer risk: a resource for clinical oncologists. J Clin Oncol 12 (8): 1724-36, 1994.8040684
Apicella C, Andrews L, Hodgson SV, et al.: Log odds of carrying an Ancestral Mutation in BRCA1 or BRCA2 for a Defined personal and family history in an Ashkenazi Jewish woman (LAMBDA). Breast Cancer Res 5 (6): R206-16, 2003.14580256
Chenevix-Trench G, Milne RL, Antoniou AC, et al.: An international initiative to identify genetic modifiers of cancer risk in BRCA1 and BRCA2 mutation carriers: the Consortium of Investigators of Modifiers of BRCA1 and BRCA2 (CIMBA). Breast Cancer Res 9 (2): 104, 2007.17466083
Hoskins KF, Stopfer JE, Calzone KA, et al.: Assessment and counseling for women with a family history of breast cancer. A guide for clinicians. JAMA 273 (7): 577-85, 1995.7837392 95139201
Adams-Campbell LL, Makambi KH, Palmer JR, et al.: Diagnostic accuracy of the Gail model in the Black Women's Health Study. Breast J 13 (4): 332-6, 2007 Jul-Aug.17593036
Fisher ER, Land SR, Fisher B, et al.: Pathologic findings from the National Surgical Adjuvant Breast and Bowel Project: twelve-year observations concerning lobular carcinoma in situ. Cancer 100 (2): 238-44, 2004.14716756
Chuba PJ, Hamre MR, Yap J, et al.: Bilateral risk for subsequent breast cancer after lobular carcinoma-in-situ: analysis of surveillance, epidemiology, and end results data. J Clin Oncol 23 (24): 5534-41, 2005.16110014
Emery J, Morris H, Goodchild R, et al.: The GRAIDS Trial: a cluster randomised controlled trial of computer decision support for the management of familial cancer risk in primary care. Br J Cancer 97 (4): 486-93, 2007.17700548

## Genetic Testing

### Factors to Consider When Offering Testing

#### Indications for testing

Experts recommend offering genetic testing when a risk assessment suggests the presence of an inherited cancer syndrome for which specific genes have been identified. The American Society of Clinical Oncology (ASCO) Policy Statement on Genetic Testing for Cancer Susceptibility proposes that genetic testing be offered when the following conditions apply:[1,2]

- An individual has a personal or family history suggestive of a genetic cancer susceptibility syndrome.
- The results of the test can be interpreted.
- Testing will influence medical management.

Characteristics used in making this determination are discussed in the PDQ summaries on the genetics of specific cancers. Even when individual and family history characteristics indicate a possible inherited cancer syndrome, individuals may elect not to proceed with testing after discussion of potential risks, benefits, and limitations, as discussed below. Conversely, individuals whose pedigrees are incomplete or uninformative due to very small family size, early deaths, or incomplete data on key family members may elect to pursue genetic testing in an attempt to better define their risk status. In these situations, it is particularly important that the pretest counseling fully explore the limitations of the testing process.

ASCO's 2010 and 2015 policy statements addressed testing for low- to moderate-penetrance genes and direct-to-consumer testing.[1,2]

ASCO’s position is that when a test, regardless of clinical utility, is ordered by a health care professional, the provider is responsible for organizing follow-up care based on the findings. For tests that are ordered by the consumer without health care professional involvement, management decisions are based on the evidence for clinical utility. For tests with accepted clinical utility, follow-up care can be guided by the evidence for cancer risk associated with the genetic test finding. However, in tests ordered by the consumer that have uncertain clinical utility, ASCO recommends that follow-up care consist of education regarding the lack of evidence regarding the test's clinical utility and that cancer risk management decisions be guided by established cancer risk factors.[1,2]

In 2015, ASCO updated its policy to address the challenges of new technologies in cancer genetics, including multigene (panel) testing for cancer genetic susceptibility, as well as incidental germline findings from somatic mutation profiling.[2] ASCO's statement supports informing patients about medically relevant germline findings discovered during somatic mutation profiling.[2]

Genetic education and counseling approaches (including the interpretation of genetic test results) will vary if genetic testing has already been attempted (for more information, see Figure 1). In general, there are two primary circumstances in which genetic testing is performed:

- Families with evidence of an inherited susceptibility that have not had any genetic testing or in which genetic testing has not identified a pathogenic variant.
- Families with a documented pathogenic variant.

Figure 1. This genetic testing algorithm depicts the multistep process of testing for cancer susceptibility.

Flowchart showing a multi-step genetic testing algorithm for testing for cancer susceptibility.

#### Value of testing an affected family member first

Genetic susceptibility testing generally yields the most useful information when a living family member with the cancer of concern is tested before other family members; this can help determine if his/her cancer has a genetic origin. If testing is deferred while follow-up with an affected relative is pending, consider providing interim cancer risk management guidelines to the unaffected proband.[3] Possible genetic testing outcomes include the following (for more information, see Figure 1):

- Pathogenic variant detected.
- No variant detected.
- Variant of uncertain significance (VUS) detected.

If a documented pathogenic variant (associated with cancer risk) is identified, risks are based on penetrance data for pathogenic variants of that specific gene. In addition, other family members may be tested for the presence or absence of this specific pathogenic variant. If no variant is found in an affected family member, testing is considered uninformative and thus there is no basis for testing unaffected relatives. Failure of the laboratory to detect a pathogenic variant in an affected family member does not rule out an inherited basis for the cancer in that family. Reasons why testing could be uninformative include the following:

- The cancer in the family may be associated with a cancer susceptibility gene other than the gene that was tested.
- The cancer in the family may be associated with a pathogenic variant, but the cancer in the specific family member who underwent testing is not associated with that variant. This can occur especially with cancers that are common in the general population, such as breast cancer or prostate cancer. The family member who is affected with the disease but is not a carrier of the pathogenic variant associated with the inherited predisposition to cancer in the family is considered a phenocopy.
- Identifying a genetic variant may not be possible given the limited sensitivity of the laboratory techniques used to detect genetic variants. There may be additional testing available to detect certain types of variants that would have been missed by the initial genetic test.
- The function of the gene could be altered by a pathogenic variant in a different gene.

Lastly, testing may reveal a VUS. This result means that a genetic variant has been found; however, the extent that this variant increases cancer risk, or whether it is associated with the history of cancer in the family, is uncertain. In this circumstance, some clues as to the significance of the variant can be derived from the following:

- The location of the variant in relation to regions and function of a gene.
- The specific change; since many variants are missense variants, not all amino acid substitutions are as significant.
- Whether the variant has been documented in the presence of a documented pathogenic variant.
- Whether the variant is associated with the branch in the family with the cancer and/or whether the variant tracks with the cancers in the family.

Unfortunately, even with this information, there is often insufficient evidence to document the significance of a specific variant, and further clarifying research is required.

If there is no close, living, affected relative to undergo testing, or the living affected relative declines testing, other options may be discussed with the patient and the testing laboratory. In rare instances, if proper authorization is secured from the family, testing the stored tissue of a deceased relative may be considered. However, genetic tests done on stored tissue are technically difficult and may not yield a definitive result. Therefore, testing an unaffected person without prior testing of an affected family member may be performed. In these instances, counseling includes discussing that a negative test result does not rule out the presence of a cancer susceptibility gene in the family or in the patient and may be uninformative.

#### Testing in families with a documented pathogenic variant

Genetic testing for a documented familial pathogenic variant can be informative and will yield one of the following results (for more information, see Figure 1):

- Positive for the familial pathogenic variant.
- Negative for the familial pathogenic variant.

If the familial pathogenic variant is detected in a family member, their cancer risks are based on penetrance data for pathogenic variants in that specific gene. If the documented pathogenic variant is not found in a family member, the risk of cancer in that individual is equivalent to cancer risk in the general population. However, other risk factors and family history from the side of the family not associated with the documented pathogenic variant may increase the cancer risk above the general population levels.

In summary, genetic education and counseling includes identifying the most informative person in the family to test, which may be an affected family member rather than the individual seeking genetic services. In addition, counseling includes a discussion of the limitations of the test, all possible test outcomes, and the consequences of identifying a VUS.[4]

#### Insurance coverage

Insurance coverage varies for cancer susceptibility testing, including multigene (panel) testing. In general, most individuals who meet specific criteria (e.g., National Comprehensive Cancer Network [NCCN] guidelines for BRCA1/BRCA2 or Lynch syndrome testing) are able to obtain insurance coverage for multigene testing.[5] Of note, some insurance companies have contracts with specific laboratories through which testing must be ordered.

The Affordable Care Act (ACA) requires that private insurers cover—with no out-of-pocket costs to the insured—genetic counseling and BRCA1/BRCA2 testing for unaffected women meeting United States Preventive Services Task Force guidelines.[6,7] Importantly, under ACA guidelines, women with a prior cancer diagnosis are not covered. The ACA does not stipulate that follow-up care based on genetic test results be covered (e.g., risk-reducing surgeries). However, some insurance companies require that pretest genetic counseling be performed by a credentialed genetics provider before testing is authorized. Before testing is ordered, it is important to verify costs and insurance coverage, including for Medicaid and Medicare patients. Medicare does not cover genetic testing if the patient has not had a cancer diagnosis associated with the pathogenic variants for which testing is ordered. In addition, unaffected individuals with Medicare are not covered for testing, even if they are tested for only a known familial pathogenic variant. Further, Medicare does not cover genetic counseling as a separately billable service.[8] For individuals without insurance coverage and the underinsured, some laboratories offer low-cost options or have financial assistance programs.

#### Genetic testing and assisted reproductive technology

There is a risk of carriers passing on cancer-associated pathogenic variants to offspring. When an individual tests positive for one pathogenic variant in a cancer susceptibility gene, counseling about reproductive implications addresses not only the risks associated with autosomal dominant inheritance but also the potential risks of having a child with two pathogenic variants in the same gene (biallelic) that could result in a severe condition.

Assisted reproductive technology can be used for preimplantation genetic testing (PGT) and for prenatal cancer predisposition genetic testing using chorionic villus sampling and amniocentesis.[9-11] For individuals with autosomal dominant cancer syndromes (e.g., those associated with APC, BRCA1/BRCA2, PTEN, or TP53 pathogenic variants), reproductive options exist for prenatal testing and PGT to detect offspring with one copy of the pathogenic variant (heterozygotes).

In some cases (e.g., carriers of germline pathogenic variants in ATM, BLM), assessing an individual’s partner's risk for carrying a pathogenic variant associated with a dominant or recessive syndrome (i.e., his or her personal and family history and ethnicity) is indicated. In the unlikely event that both parents are heterozygous for specific pathogenic variants, there is a 25% risk that a child will be homozygous and could have a severe phenotype. In light of this information, couples may consider PGT or prenatal testing.

A proposed analytic framework for counseling carriers about reproduction options includes consideration of the following issues:[10]

1. Does the cancer syndrome include childhood malignancies or significant morbidity or mortality at an early age?
2. What is the penetrance associated with the genetic variant?
3. How severe is the syndrome phenotype?
4. Are there interventions available that decrease the pathogenic variant-associated cancer risk or are proven to detect cancer early when it is in a treatable form?
5. Is there evidence of a different phenotype if an individual is a heterozygous or homozygous carrier?[12,13]

In a study of 320 patients with different hereditary cancer syndromes, most were unaware of PGT; however, the majority expressed interest in learning more about the availability of PGT.[14] Patients also preferred having a discussion about PGT with their genetic counselor or primary physician. Disease-specific factors (e.g., severity of the hereditary condition, quality of life, and medical interventions) and individual factors (e.g., gender, childbearing status, and religious beliefs) affected patient attitudes about PGT.

### Determining the Test to Be Used

Genetic testing is highly specialized. There are also multiple molecular testing methods available, each with its own indications, costs, strengths, and weaknesses. Depending on the method employed and the extent of the analysis, different tests for the same gene will have varying levels of sensitivity and specificity. Even assuming high analytic validity, genetic heterogeneity makes test selection challenging. Several different genetic syndromes may underlie the development of a particular cancer type. For example, hereditary colorectal cancer may be due to familial adenomatous polyposis (FAP), Lynch syndrome, Peutz-Jeghers syndrome, juvenile polyposis syndrome, or other syndromes. Each of these has a different genetic basis. In addition, different genes may be responsible for the same condition (e.g., Lynch syndrome can be caused by pathogenic variants in one of several mismatch repair [MMR] genes).

In some genes, the same pathogenic variant has been found in multiple, apparently unrelated families. This observation is consistent with a founder effect, wherein a pathogenic variant identified in a contemporary population can be traced back to a small group of founders isolated by geographic, cultural, or other factors. For example, two specific BRCA1 pathogenic variants (68_69delAG and 5266dup, also known in the literature as 185delAG and 5382insC) and one BRCA2 pathogenic variant (5946delT, also known as 6174delT) have been reported to be common in Ashkenazi Jews. Other genes also have reported founder pathogenic variants. The presence of founder pathogenic variants has practical implications for genetic testing. Many laboratories offer directed testing specifically for ethnic-specific alleles. This greatly simplifies the technical aspects of the test but is not without limitations. For example, approximately 15% of BRCA1 and BRCA2 pathogenic variants that occur among Ashkenazim are nonfounder pathogenic variants.[15] Also, for genes in which large genome rearrangements are common in the founder population, ordering additional testing using different techniques may be needed.

Allelic heterogeneity (i.e., different variants within the same gene) can confer different risks or be associated with a different phenotype. For example, though the general rule is that adenomatous polyposis coli (APC) pathogenic variants are associated with hundreds or thousands of colonic polyps and colon cancer of the classical FAP syndrome, some APC pathogenic variants cause a milder clinical picture, with fewer polyps and lower colorectal cancer risk.[16,17] In addition, other disorders may be part of the FAP spectrum. Pathogenic variants in a certain portion of the APC gene also predispose to retinal changes, for example, when pathogenic variants in a different region of APC predispose to desmoid tumors.

Since hereditary cancer syndromes can have varying presentations and overlapping phenotypes, selecting the appropriate genetic test may require knowledge on the following topics:

- Genetic syndromes.
- Diagnostic methods used for identifying pathogenic variants.
- Correlations between clinical and molecular test findings.
- Information regarding rapidly changing genetic testing options.

See the following summaries for more information:

- Genetics of Breast and Gynecologic Cancers
- Genetics of Colorectal Cancer
- Genetics of Endocrine and Neuroendocrine Neoplasias
- Genetics of Skin Cancer
- Genetics of Renal Cell Carcinoma
- Genetics of Prostate Cancer

#### Multigene (panel) testing

Next-generation sequencing (NGS) and the removal of most patent barriers to diagnostic DNA sequencing [18] have resulted in the availability of multigene testing, which can simultaneously test more than 50 genes for pathogenic variants, often at costs comparable to single-gene testing. These multigene panels can include genes with pathogenic variants that are associated with high risks of cancer and genes that confer moderate and uncertain risks. The multigene panels can be limited to specific cancer types (e.g., breast, ovarian, colon) or can include many cancer types. This type of testing has both advantages and disadvantages, and much of the information presented in this section is not based on empirical data but rather on commentaries.

##### Genetic education and counseling for multigene testing

ASCO has stressed the importance of genetic counseling to ensure patients are adequately informed about the implications of this type of testing and recommends that tests be ordered by cancer genetic professionals.[2,19] Yet, the use of multigene testing requires modification of traditional approaches to genetic counseling.[20,21] Optimal evidence-based counseling strategies have not yet been established. Unlike in-person, single-gene pretest genetic counseling models, these approaches have not been examined for outcomes of counseling such as comprehension, satisfaction, psychosocial outcomes, and testing uptake. Table 1 summarizes recommendations from ASCO on elements of pretest genetic counseling and informed consent for germline cancer genetic testing.[2]

Table 1. Elements of Pretest Genetic Counseling and Informed Consent for Germline Cancer Genetic Testing^a^

Topic | Traditional Germline Cancer Genetic Testing | Multigene Panel Germline Cancer Genetic Testing
Gene Information | Specific gene(s) or gene variant(s) being tested. | Review of specific genes included in a multigene panel may need to be batched because it is not feasible to individually cover each gene.
Gene Information | Risks associated with the gene(s) or gene variants(s) and implications for health care. | Describe high-penetrance gene(s) and/or syndromes included in the multigene panel (i.e., hereditary breast-ovarian syndrome, Lynch syndrome, hereditary diffuse gastric cancer, Li-Fraumeni syndrome), possible detection based on personal and family history and general implications for health care.
Gene Information | Risks associated with the gene(s) or gene variants(s) and implications for health care. | Describe generally genes of uncertain clinical utility.
Possible Test Outcomes | • Pathogenic variant detected.
Possible Test Outcomes | • No variant detected.
Possible Test Outcomes | • Variant of uncertain significance (VUS) detected.
Possible Test Outcomes | | Variant in a gene for which there is:
Possible Test Outcomes | | • Limited evidence regarding penetrance.
Possible Test Outcomes | | • Discordant findings (pathogenic variant identified in a gene that is inconsistent with the patient's personal and/or family history).
Possible Test Outcomes | | Increased rate of VUS.
Risks, Benefits, and Limitations of Genetic Testing | Psychosocial implications of test results.
Risks, Benefits, and Limitations of Genetic Testing | Confidentiality considerations, including privacy, data security, and placement of results (i.e., electronic health record).
Risks, Benefits, and Limitations of Genetic Testing | Use of DNA sample(s) for future research.
Risks, Benefits, and Limitations of Genetic Testing | Employment and insurance discrimination risks and protections.
Risks, Benefits, and Limitations of Genetic Testing | Costs involved in testing and scope of insurance coverage if applicable.
Risks, Benefits, and Limitations of Genetic Testing | Whether the genetic health care professional is employed by the testing company.
Implications of Genetic Testing for Family Members | Pattern of variant transmission and risks of inheritance in children and other family members.
Implications of Genetic Testing for Family Members | Importance of sharing test results with family members.
Implications of Genetic Testing for Family Members | Possible reproductive implications associated with pathogenic variants in genes associated with recessive conditions (i.e., ATM, Fanconi anemia [BRCA2, PALB2], NBN, BLM).
Use of Genetic Test Results | Implications of genetic test results on health care.

^a^Adapted from Robson et al.[2]

##### Research examining multigene testing

The range of results from NGS multigene panels is emerging in both data from clinical and laboratory series. Several of the studies are collaborations between the two. There are several important caveats about the research that has been conducted so far regarding multigene testing:

- The studies differ in their aims, approaches, ascertainment of subjects, and panels used.
- Laboratory- and clinic-based studies likely differ regarding their sampling frames (the population a study draws from and its characteristics). For example, some studies may include testing by a wide variety of health care professionals, some of whom may not be as experienced in triaging, testing, and advising high-risk patients.[22]
- Testing methodologies also differ among laboratories regarding exon/intron coverage, read depth, Sanger sequencing confirmation, and variant interpretation.[23]
- The genes to be tested as part of a multigene panel are constantly changing. In some studies, the composition of multigene panels changed during the course of the study, usually to include more genes.[24]
- Some patient populations included a mix of patients already tested by traditional single-gene methods and those undergoing testing for the first time, making it difficult to establish true diagnostic yield.[25,26]
- In the studies that replicated previous BRCA testing with a panel, the analytic validity of the NGS multigene panel tests is equivalent to the former single-gene tests, with almost 100% concordance in patients who had both single-gene BRCA testing and multigene testing.[25,26]

In high-risk individuals who meet criteria for hereditary cancer genetic testing but in whom no pathogenic variant was identified from single-gene testing, panel testing may identify other clinically actionable variants.[27,28] For example, the additional yield of multigene testing in individuals in whom a BRCA1/BRCA2 pathogenic variant was not detected currently seems to be approximately 4%.[26,29,30] The most common non-BRCA pathogenic variants found are in CHEK2, ATM, and PALB2.[26,29-31] In some cases, the identification of pathogenic variants from panel testing resulted in additional recommendations for screening and risk reduction beyond what would have been indicated based on family history alone.[30,32-34]

Selected reports from 2014 to 2018, which included 1,000 to 10,000 tested individuals, showed variation in pathogenic variant and VUS rates.[23,24,26,30,35-38] Pathogenic variant rates ranged from 7% to 14%; VUS rates ranged from 19% to 41% and increased with the number of genes included on the panel, but decreased in the later studies, likely because of larger data pools and refinements in variant interpretation. Additionally, VUS rates were higher in non-White individuals, likely because of the limited availability of test result data needed for accurate determination of risk.[38]

A large study published by a commercial laboratory included more than 252,000 individuals who were tested with a 25-gene panel between 2013 and 2016.[39] The study population did not have prior cancer genetic testing, 97% were female, and 93% met NCCN criteria for hereditary breast and ovarian cancer (HBOC) or Lynch syndrome testing. Half of the pathogenic variants found for HBOC or Lynch syndrome were not in the expected genes associated with these syndromes (BRCA1, BRCA2, MLH1, MSH2, MSH6, and PMS2).

##### Outcomes of multigene testing

Results from multigene tests have several possible outcomes, including the following:[19]

- No variant detected.
- VUS detected.
- Pathogenic variant in a high-penetrance gene concordant with the existing personal/family history (e.g., a germline MSH2 pathogenic variant in an individual who meets Amsterdam criteria for Lynch syndrome).
- Pathogenic variant in a high-penetrance gene discordant with the existing personal/family history (e.g., a germline CDH1 pathogenic variant in an individual with no personal/family history of gastric cancer).
- Pathogenic variant in a moderate-penetrance gene (e.g., CHEK2, ATM).
- Pathogenic variant in a gene with uncertain cancer risks and/or cancer associations.

Results can also reveal more than one finding given that multiple genes are being tested simultaneously and the elevated rate of VUS.[21] Rates of both VUS and pathogenic variants vary across different racial and ethnic groups.[40]

##### Considerations when using multigene testing

Using multigene panels can be complex. However, this approach may offer advantages over sequential testing strategies. For example, in some types of cancer, several genes can be associated with specific phenotypes; therefore, testing for all genes associated with a given phenotype can save both time and money.[41] Additionally, multigene panel testing may identify the genetic basis of cancer in families with the following: a differential diagnosis list that includes multiple syndromes, or a family history that does not meet genetic testing criteria for a hereditary cancer syndrome.[21,41] For more information on factors that make family history difficult to interpret, see the Analysis of the family history section.

However, there can be challenges when employing this testing approach. Clinical laboratories now offer a varying array of clinical cancer susceptibility gene panels.[42,43] Multigene panels continue to evolve, and the genes included on the panels can change. Other challenges of interpreting multigene test results include higher rates of VUS than those seen in single-gene testing (the rate of VUS increases with the number of genes tested),[24] higher rates of VUS in some racial and ethnic minority populations,[32,40,44] and the detection of variants in genes associated with uncertain cancer risks.

Providers who determine a patient's genetic testing strategy may also consider these additional challenges: the patient's out-of-pocket and overall expenses, insurance reimbursement for the genetic test, the genetic test's turn-around-time, ease of ordering the genetic test from a laboratory, the probability of identifying a VUS and managing this finding (via VUS reclassification and access to additional variant data), technical differences between genetic tests (such as the presence of a deletion/duplication assay), patient preference, and a patient's clinical history.[2,41,42,45]

Practice guidelines for optimal clinical use of multigene tests continue to evolve.[2,46] The NCCN and ASCO guidelines suggest that multigene panel testing may be more efficient when there are multiple cancer syndromes or genes on the differential diagnosis list.[2,46]

Another important consideration is that multigene tests may include genes in which pathogenic variants are associated with moderate or uncertain penetrance. Management of individuals with pathogenic variants in such genes can present additional challenges, particularly when expert consensus or evidence-based recommendations are not available. For more information on moderate- and low-penetrance, see Figure 1 in Cancer Genetics Overview. Moreover, there may be limited or no evidence to support changes to medical management based on the level of risk or uncertain risk; however, management may still be affected by family history.[1,2] A framework for clinical management incorporates emerging data on age-specific, lifetime, and absolute cancer risks conferred by pathogenic variants in several moderate-risk genes.[47] For more information about frameworks for clinical management, see the Penetrance of Inherited Susceptibility to Hereditary Breast and/or Gynecologic Cancers section in Genetics of Breast and Gynecologic Cancers.

#### Regulation of genetic tests

Government regulation of genetic tests to date remains extremely limited in terms of both analytic and clinical validity with little interagency coordination.[48] The Centers for Medicare & Medicaid Services, using the Clinical Laboratory Improvement Act (https://www.cms.gov/Regulations-and-Guidance/Legislation/CLIA/index?redirect=/CLIA/09_CLIA_Regulations_and_Federal_Register_Documents.asp#TopOfPage) (CLIA), regulates all clinical human laboratory testing performed in the United States for the purposes of generating diagnostic or other health information. CLIA regulations address personnel qualifications, laboratory quality assurance standards, and documentation and validation of tests and procedures.[49] For laboratory tests themselves, CLIA categorizes tests based on the level of complexity into waived tests, moderate complexity, or high complexity. Genetic tests are considered high complexity, which indicates that a high degree of knowledge and skill is required to perform or interpret the test. Laboratories conducting high complexity tests must undergo proficiency testing at specified intervals, which consists of an external review of the laboratory's ability to accurately perform and interpret the test.[48,50] However, a specialty area specific for molecular and biologic genetic tests has yet to be established; therefore, specific proficiency testing of genetic testing laboratories is not required by CLIA.[48]

In regard to analytic validity, genetic tests fall into two primary categories; test kits and laboratory-developed tests (previously called home brews). Test kits are manufactured for use in laboratories performing the test and include all the reagents necessary to complete the analysis, instructions, performance outcomes, and details about which genetic variants can be detected. The U.S. Food and Drug Administration (FDA) regulates test kits as medical devices; however, despite more than 1,000 available genetic tests, there are fewer than ten FDA-approved test kits.[50] Laboratory-developed tests are performed in a laboratory that assembles its own testing materials in-house;[50] this category represents the most common form of genetic testing. Laboratory-developed tests are subject to the least amount of oversight, as neither CLIA nor the FDA evaluate the laboratories' proficiency in performing the test or clinical validity relative to the accuracy of the test to predict a clinical outcome.[48,50] The FDA does regulate manufactured analyte-specific reagents (ASRs) as medical devices. These small molecules are used to conduct laboratory-developed tests but can also be made by the laboratory. ASRs made in the laboratory are not subject to FDA oversight. For laboratory-developed tests utilizing manufactured commercially available ASRs, the FDA requires that the test be ordered by a health professional or other individual authorized to order the test by state law. However, this regulation does not distinguish between health providers caring for the patient or health providers who work for the laboratory offering the test.[50]

In addition to the regulation of classical clinical genetic tests is the regulatory oversight of research genetic testing. Laboratories performing genetic testing on a research basis are exempt from CLIA oversight if the laboratory does not report patient-specific results for the diagnosis, prevention, or treatment of any disease or impairment or the assessment of the health of individual patients.[48] However, there are anecdotal reports of research laboratories providing test results for clinical purposes with the caveat that the laboratory recommends that testing be repeated in a clinical CLIA-approved laboratory. In addition, there is no established mechanism that determines when a test has sufficient analytic and clinical validity to be offered clinically.[50] Currently, the decision to offer a genetic test clinically is at the discretion of the laboratory director.

Evidence regarding the implications of this narrow regulatory oversight of genetic tests is limited and consists predominantly of laboratory director responses to quality assurance surveys. A survey of 133 laboratory directors performing genetic tests found that 88% of laboratories employed one or more American Board of Medical Genetics (ABMG)-certified or ABMG-eligible professional geneticists, and 23% had an affiliation with at least one doctoral-prepared geneticist. Eight percent of laboratories did not employ and were not affiliated with doctoral-level genetics professionals. Laboratory-developed tests were performed in 70% of laboratories. Sixty-three percent of laboratories provided an interpretation of the test result as part of the test report.[51] Another survey of 190 laboratory directors found that 97% were CLIA-certified for high complexity testing. Sixteen percent of laboratories reported no specialty area certification; those without specialty certification represented laboratories with the most volume of tests performed and offered the most extensive test selection.[48] Of laboratories with specialty certification, not all had certification relevant to genetic tests, with 48% reporting pathology certification, 46% chemistry certification, and 41% clinical cytogenetics certification. Sixteen percent of directors reported participation in no formal external proficiency testing program, although 77% performed some informal proficiency testing when a formal external proficiency testing program was not available.

The most frequent reason cited for lack of proficiency testing participation was lack of available proficiency testing programs. Laboratory directors estimated that in the past 2 years 37% issued three or fewer incorrect reports, and 35% issued at least four incorrect reports. Analytic errors such as faulty reagent, equipment failure, or human error, increased 40% with each decrease in level of proficiency training completed.[48] An international genetic testing laboratory director survey involving 18 countries found that 64% of the 827 laboratories that responded accepted samples from outside their country.[52] Similar to the U.S. study, 74% reported participation in some form of proficiency testing. Fifty-three percent of the laboratories required a copy of the consent to perform the test, and 72% of laboratories retained specimens indefinitely that were submitted for testing.[52]

The U.S. Department of Health and Human Services Secretary’s Advisory Committee on Genetics, Health, and Society has published a detailed report regarding the adequacy and transparency of the current oversight system for genetic testing in the United States.[53] The Committee identified gaps in the following areas:

- Regulations governing clinical laboratory quality.
- Oversight of the clinical validity of genetic tests.
- The number and identification of laboratories performing genetic tests and the specific genetic tests being performed.
- Level of current knowledge about the clinical usefulness of genetic tests.
- Educational preparation in genetics of health providers, the public health community, patients, and consumers.

In October 2014, the FDA posted the notification regarding its plans to develop draft guidance on the regulation of laboratory-developed tests.[54] Draft guidance documents outlining the framework for regulatory oversight for the industry and clinical laboratories were published later in 2014 for public review and comment. Given the potential of such regulatory action to affect the wide spectrum of genetic tests in clinical practice, proposed draft guidelines have been discussed and reviewed by a number of professional associations, eliciting policy statements and analyses from various professional associations, including the American Society of Human Genetics (ASHG) (https://www.ashg.org/wp-content/uploads/2015/02/PS-201502.pdf) and the Association for Molecular Pathology (https://www.amp.org/AMP/assets/File/position-statements/2015/AMPResponseFDACaseReportFinal.pdf?pass=48?). The issue of FDA oversight of laboratory-developed tests remains under consideration.

### Direct-to-Consumer (DTC) Genetic Tests

Most genetic testing for cancer and other health risks is offered by health care providers based on a patient’s personal history, family history, or ethnicity. Increasingly, however, individuals can order genetic testing through DTC companies without the input of health care providers. DTC tests may provide information about ancestry, paternity, propensity toward certain physical traits, risk of adverse drug reactions, and disease risks.

#### Genotyping for carrier status and disease risks

In 2015, the FDA provided clearance (https://wayback.archive-it.org/7993/20170722112110/https://www.fda.gov/NewsEvents/Newsroom/PressAnnouncements/ucm435003.htm) for a large DTC company (23andMe) to market carrier screening for Bloom syndrome, which is associated with increased cancer risks in homozygotes as well as other phenotypic features. Subsequently, DTC carrier testing for several conditions became available. In 2017, the FDA allowed 23andMe to market DTC tests for ten diseases or conditions including late-onset Alzheimer disease, Parkinson disease, and hereditary thrombophilia.[55] It is important to note that the carrier and health tests authorized for marketing by the FDA are performed by genotyping, which means that only specific nucleotides or bases are targeted for analysis; sequencing is not performed.[56] Thus, while the false-positive or false-negative rate for a specific genotype is very low (i.e., analytic validity is high), other pathogenic variants are not analyzed, nor is the entire sequence of the gene. Thus, the false-negative rate due to untested pathogenic variants as well as other gene abnormalities is high.

#### Genotyping for pathogenic variants in BRCA1 and BRCA2

In 2023, the FDA authorized 23andMe to market a test that included 44 pathogenic variants in BRCA1 and BRCA2, including the three BRCA1 and BRCA2 founder pathogenic variants that are commonly identified in individuals of Ashkenazi Jewish descent.[57,58]

It is crucial for individuals who obtain a BRCA1/BRCA2 (or any health-related) positive result from DTC testing to pursue clinical confirmation of such a result. Clinical confirmation entails repeating the test in a CLIA-certified laboratory (https://www.cms.gov/Regulations-and-Guidance/Legislation/CLIA/index?redirect=/CLIA/09_CLIA_Regulations_and_Federal_Register_Documents.asp#TopOfPage), as well as individual review and verification of the result by laboratory personnel.

A potential advantage of DTC testing of these BRCA1/BRCA2 pathogenic variants is that it will identify individuals who would not have been otherwise aware of their increased risk of associated cancers, for example if they have no personal or family history of breast, ovarian, or prostate cancer. This is one of the main arguments for population-based screening for BRCA1/BRCA2 pathogenic variants.

However, a negative result does not rule out other hereditary factors or account for other clinical indicators, genetic and nongenetic, of increased cancer risk. Thus, for most individuals who test negative for the three BRCA1/BRCA2 variants, the results do not provide reassurance about their cancer risks.[59] For high-risk individuals in particular (i.e., those with a history suggestive of hereditary breast/ovarian cancer) a negative result from this limited testing is incomplete, given that it does not assess the presence or absence of other pathogenic variants in BRCA1/BRCA2 or in many other cancer-associated genes.

#### Consumer-directed clinical testing

Consumer-directed clinical testing is used to describe a hybrid approach to genetic testing, whereupon clinical–grade genetic testing can be initiated and selected by a consumer; however, an authorized provider (e.g., primary care physician, nurse practitioner, or genetic counselor) is required to order the test.[60] The test ordering may be coordinated by the testing company. Genetic counseling may also be offered by the laboratory to explain the results.

With respect to cancer genetic testing, there are clinical, CLIA-certified laboratories that offer multigene (panel) tests as a consumer-directed service.[61] Factors to consider when genetic testing is ordered this way include:

1. Is the test the same as what would have been ordered by the individual’s own health care provider after review of personal and family history?
  Multigene (panel) tests may not include all high- to moderate-risk genes in the differential, or newer/preliminary evidence genes.
2. Are variants of uncertain significance (VUS) reported back to the consumer, and if so, is the individual re-contacted if the VUS is reclassified?
  This is an important question to ask before testing is performed.
3. What is the cost of testing?
  Particularly for individuals who meet criteria for testing, insurance may cover the cost, whereas the consumer is responsible for the costs of consumer-directed testing. However, for individuals who do not meet criteria for testing and/or for whom insurance will not pay, the cost of consumer-directed testing may not be higher than out-of-pocket costs when ordered after pretest genetic counseling.
  Some insurance companies require patients to have pretest genetic counseling by a credentialed genetics provider (and to meet specific eligibility criteria) for the testing to be covered. Consumer-directed testing thus eliminates the need for this requirement.

#### Testing for single nucleotide variants (SNVs)

DTC companies offer SNV-based testing to generate information about health risks, including risks of cancer. Selection of SNVs may be based on data from genome-wide association studies (GWAS). However, there is no validated algorithm outlining how to generate cancer risk estimates from different SNVs, which individually are generally associated with moderately increased disease risks (usually conferring odds ratios <2.0) or modestly decreased disease risks.[62] For more information, see the GWAS section in Cancer Genetics Overview. As a result, predicted disease risks from different DTC companies may yield different results.

Multiple studies have found that SNV testing has not been validated as an accurate risk assessment tool. Hence, SNVs cannot replace the collection, integration, and interpretation of personal/family history risk factor information by qualified health care professionals.[63-68] However, studies are aiming to better understand the clinical applications of SNV testing.[69-71] For more information about polygenic risk scores, see the Polygenic risk scores for breast and ovarian cancer section in Genetics of Breast and Gynecologic Cancers, the Genetic Polymorphisms and CRC Risk section in Genetics of Colorectal Cancer, and the Common Risk Variants and Polygenic Risk Scores for Prostate Cancer section in Genetics of Prostate Cancer.

#### DTC whole-exome/genome sequencing and interpretation

DTC testing companies offer whole-genome sequencing (WGS) or whole-exome sequencing (WES), including SNV data. For more information about WGS and WES, see the Clinical Sequencing section in Cancer Genetics Overview. Consumers who submit their DNA to a DTC lab may have access to their raw sequence data and may consult with other companies, websites, and open-access databases for interpretation.[72,73] However, these data must be interpreted with caution. A clinical lab found that 40% of variants reported in DTC raw data were false positives (i.e., low analytic validity because the identified variant was not present).[74] In addition, variants designated as increased risk in the raw data were classified as benign by clinical laboratories and public databases.[74] This misinterpretation can lead to unnecessary medical procedures/testing and underscores the importance of clinically confirming all potentially medically actionable genetic variants identified by DTC testing.

The following are factors to consider when determining the accuracy of DTC testing and the utility of its sequence data for cancer (or other disease) risk assessment: the sequencing depth of the genes of interest, if large rearrangements or gene deletions can be detected, and if/how positive results are confirmed (e.g., through Sanger sequencing). For example, if sequencing depth is low or rare variants cannot be detected, false-negative results may be a concern. DTC testing may also call DNA sequence changes pathogenic when confirmatory testing would identify these variants as benign (false positive). When WES or WGS is performed, VUS will likely be identified,[75] and DTC companies have varying protocols for VUS classification (these protocols may not be consistent with national guidelines).[76] As evidence evolves and variants are reclassified, consumers must understand how DTC labs update information, if at all, and if these labs will re-contact them with revised interpretations.

#### Considerations

There may be potential benefits associated with DTC testing. DTC marketing and provision of genetic tests may promote patient autonomy.[63] Individuals may develop an increased awareness of the importance of family history, the relationship between risk and family history, the role of genetics in disease, and a better understanding of the value of genetic counseling.[77] Although results of SNV-based DTC testing appear to motivate some individuals to seek the advice of their doctor, make lifestyle changes, and pursue screening tests,[78-81] short-term modest effects on risk perception after notification of an elevated risk (e.g., for cancer) may not significantly alter lifestyle or cancer screening behaviors.[82,83] Further, psychological distress has not been widely reported among consumers who have undergone DTC testing for a variety of conditions.[80] However, little is known about how individuals respond after learning that they carry pathogenic variants in high-risk genes such as BRCA1/BRCA2 when testing is performed within a DTC context and without traditional forms of pre- and posttest genetic education and counseling.

Given the complexity of genomic testing, several professional organizations have released position statements about DTC genetic testing. For example, in 2010, ASCO published a position statement outlining several considerations related to DTC cancer genomic tests, including those mentioned above.[1] They endorsed pre- and posttest genetic counseling and informed consent by qualified health care professionals. ASCO’s 2015 position statement on genetic and genomic testing for cancer susceptibility reinforces the importance of provider education given the complexity of genomic testing and interpretation and discusses their recommendations for regulatory review of genomic tests, including those offered by DTC companies.[2]

In 2016, a statement by the American College of Medical Genetics and Genomics about DTC genetic testing similarly endorsed the involvement of qualified genetics professionals in the processes of test ordering and interpretation.[84] The statement also emphasized the need to incorporate established methods of risk assessment into disease risk prediction (such as personal and family medical history information) and stressed that consumers need to be informed about the potential limitations and risks associated with DTC testing.[85]

### Informed Consent

Informed consent can enhance preparedness for testing, including careful weighing of benefits and limitations of testing, minimization of adverse psychosocial outcomes, appropriate use of medical options, and a strengthened provider-patient relationship based on honesty, support, and trust.

Consensus exists among experts that a process of informed consent should be an integral part of the pretest counseling process.[86] This view is driven by several ethical dilemmas that can arise in genetic susceptibility testing. The most cited concern is the possibility of insurance or employment discrimination if a test result, or even the fact that an individual has sought or is seeking testing, is disclosed. In 2008, Congress passed the Genetic Information Nondiscrimination Act of 2008 (GINA). This federal law provides protections related to health insurance and employment discrimination based on genetic information. However, GINA does not cover life, disability, or long-term-care insurance discrimination.[87] For more information, see the GINA section. A related issue involves stigmatization that may occur when an individual who may never develop the condition in question, or may not do so for decades, receives genetic information and is labeled or labels himself or herself as ill. Finally, in the case of genetic testing, medical information given to one individual has immediate implications for biological relatives. These implications include not only the medical risks but also disruptions in familial relationships. The possibility for coercion exists when one family member wants to be tested but, to do so optimally, must first obtain genetic material or information from other family members.

Inclusion of an informed consent process in counseling can facilitate patient autonomy.[88] It may also reduce the potential for misunderstanding between patient and provider. Many clinical programs provide opportunities for individuals to review their informed consent during the genetic testing and counseling process. Initial informed consent provides a verbal and/or written overview of the process.

Some programs use a second informed consent process before disclosure to the individual of his or her genetic test results. This process allows for the possibility that a person may change his or her mind about receiving test results. After the test result has been disclosed, a third informed consent discussion often occurs. This discussion concerns issues regarding sharing the genetic test result with health providers and/or interested family members, currently or in the future. Obtaining written permission to provide the test result to others in the family who are at risk can avoid vexing problems in the future should the individual not be available to release his or her results.

#### Core elements of informed consent

Major elements of an informed consent discussion are highlighted in the preceding section. The critical elements, as described in the literature,[1,2,89,90] include the following:

- Specific test being performed.
- Elicitation and discussion of a person’s expectations, beliefs, goals, and motivations.
- Explanation of how inheritance of genetic factors may affect cancer susceptibility.
- Clarification of a person’s increased risk status.
- Discussion of potential benefits, risks, and limitations of testing.
- Discussion of costs and logistics of testing and follow-up.
- Discussion of possible outcomes of testing (e.g., true positive, true negative, VUS, inconclusive, false positive, false negative, secondary findings).
- Discussion of medical management options based on risk assessment and/or test results available for those who choose to test, for those who choose not to test, and for those who have positive, negative, or inconclusive results.
- Data on efficacy of methods of cancer prevention and early detection.
- Discussion of possible psychological, social, economic, and family dynamic ramifications of testing or not testing.
- Discussion of a genetic test result's implications for family members; patients may be asked to inform their family member(s) about their genetic test results.[91]
- Discussion of alternatives to genetic testing (e.g., tissue banking, risk assessment without genetic testing).
- Attainment of verbal and written informed consent or clarification of the decision to decline testing.

All individuals considering genetic testing should be informed that they have several options even after the genetic testing has been completed. They may decide to receive the results at the posttest meeting, delay result notification, or less commonly, not receive the results of testing. They should be informed that their interest in receiving results will be addressed at the beginning of the posttest meeting and that time will be available to review their concerns and thoughts on notification. It is important that individuals receive this information during the pretest counseling to ensure added comfort with the decision to decline or defer result notification even when test results become available.

#### Testing in children

Genetic testing for pathogenic variants in cancer susceptibility genes in children is particularly complex. While both parents [92] and providers [93] may request or recommend testing for minor children, many experts recommend that unless there is evidence that the test result will influence the medical management of the child or adolescent, genetic testing should be deferred until legal adulthood (age 18 y or older) because of concerns about autonomy, potential discrimination, and possible psychosocial effects.[94-96] A number of cancer syndromes include childhood disease risk, such as retinoblastoma, multiple endocrine neoplasia (MEN) types 1 and 2 (MEN1 and MEN2), neurofibromatosis types 1 and 2 (NF1 and NF2), Beckwith–Wiedemann syndrome, Fanconi anemia, FAP, and Von Hippel-Lindau disease (VHL).[97,98] As a consequence, decisions about genetic testing in children are made in the context of a specific gene in which a pathogenic variant is suspected. The ASCO statement on genetic testing for cancer susceptibility maintains that the decision to consider offering childhood genetic testing should take into account not only the risk of childhood malignancy but also the evidence associated with risk-reduction interventions for that disorder.[1] Specifically, ASCO recommends that:

- When screening or preventive strategies during childhood are available (e.g., MEN and FAP), testing should be encouraged on clinical grounds.
- When no risk reduction strategies are available in childhood and the probability of developing a malignancy during childhood is very low (e.g., hereditary breast/ovarian cancer syndrome), testing should not be offered.
- Some patients may be at risk of developing a malignancy during childhood without the availability of validated risk-reduction strategies (e.g., TP53 pathogenic variants). The decision to test in such circumstances is particularly controversial.[1]

Special considerations are required when genetic counseling and testing for pathogenic variants in cancer susceptibility genes are considered in children. The first issue is the age of the child. Young children, especially those younger than 10 years, may not be involved or may have limited involvement in the decision to be tested, and some may not participate in the genetic counseling process. In these cases, the child’s parents or other legal surrogate will be involved in the genetic counseling and will ultimately be responsible for making the decision to proceed with testing.[1,99] Counseling under these circumstances incorporates a discussion of how test results will be shared with the child when he or she is older.[1] Children aged 10 to 17 years may have more involvement in the decision-making process.[100] In a qualitative study of parents and children aged 10 to 17 years assessing decision making for genetic research participation, older, more mature children and families with open communication styles were more likely to have joint decision making. Most children in this study felt that they should have the right to make the final decision for genetic research participation, although many would seek input from their parents.[100] While this study is specific to genetic research participation, the findings allude to the importance children aged 10 to 17 years place on personal decision making regarding factors that impact them. Unfortunately cognitive and psychosocial development may not consistently correlate with the age of the child.[99] Therefore, careful assessment of the child’s developmental stage may help in the genetic counseling and testing process to facilitate parent and child adaptation to the test results. Another complicating factor includes potential risks of discrimination. For more information, see the Employment and Insurance Discrimination section.

The consequences of genetic testing in children have been reviewed.[99] In contrast to observations in adults, young children in particular are vulnerable to changes in parent and child bonding based on test results. Genetic testing could interfere with the development of self-concept and self-esteem. Children may also be at risk of developing feelings of survivor guilt or heightened anxiety. All children are especially susceptible to not understanding the testing, results, or implications for their health. As children mature, they begin to have decreased dependency on their parents while developing their personal identity. This can be altered in the setting of a serious health condition or an inherited disorder. Older children are beginning to mature physically and develop intimate relationships while also changing their idealized view of their parents. All of this can be influenced by the results of a genetic test.[99] In its recommendations for genetic testing in asymptomatic minors, the European Society of Human Genetics emphasizes that parents have a responsibility to inform their children about their genetic risk and to communicate this information in a way that is tailored to the child’s age and developmental level.[101,102]

In summary, genetic testing may be considered in children if the results may alter the child's medical treatment and positively impact his/her health outcomes. Deferral of genetic testing is suggested when the risk of childhood malignancy is low or absent and/or there is no evidence that interventions can reduce risk.[1] When genetic testing is offered to a child, the child’s developmental stage is used to determine his/her involvement and who has legal authority to provide consent. It is important for providers to understand a family's psychosocial state and dynamics regarding potential genetic test results; this will enable the provider to give appropriate support when disclosing the child's genetic test result.

For more information about testing children for hereditary cancer syndromes, see the following summaries:

- Genetics of Breast and Gynecologic Cancers
- Genetics of Colorectal Cancer
- Multiple Endocrine Neoplasia Type 2

#### Testing in vulnerable populations

Genetic counseling and testing require special considerations when used in vulnerable populations. In 1995, the American Society of Human Genetics published a position statement on the ethical, legal, and psychosocial implications of genetic testing in children and adolescents as a vulnerable population.[95] However, vulnerable populations encompass more than just children. Federal policy applicable to research involving human subjects, 45 CFR Code of Federal Regulations part 46 Protection Of Human Subjects (https://www.hhs.gov/ohrp/regulations-and-policy/regulations/45-cfr-46/index.html), considers the following groups as potentially vulnerable populations: prisoners, traumatized and comatose patients, terminally ill patients, older individuals who are cognitively impaired and/or institutionalized, ethnic minorities, students, employees, and individuals from outside the United States. Specific to genetic testing, the International Society of Nurses in Genetics (https://www.isong.org/resources/Documents/PS_Genetic_Counseling.pdf) further expanded the definition of vulnerable populations to also include individuals with hearing and language deficits or conditions limiting communication (for example, language differences and concerns with reliable translation), cognitive impairment, psychiatric disturbances, clients undergoing stress due to a family situation, those without financial resources, clients with acute or chronic illness and in end-of-life, and those in whom medication may impair reasoning.

Genetic counseling and testing in vulnerable populations raise special considerations. The aim of genetic counseling is to help people understand and adapt to the medical, psychological, and familial implications of genetic contributions to disease, which in part involves the meaningful exchange of factual information.[103] In a vulnerable population, health care providers need to be sensitive to factors that can impact the ability of the individual to comprehend the information. In particular, in circumstances of cognitive impairment or intellectual disability, special attention is paid to whether the individual’s legally authorized representative should be involved in the counseling, informed consent, and testing process.

Providers need to assess all patients for their ability to make an uncoerced, autonomous, informed decision before proceeding with genetic testing. Populations that do not seem vulnerable (e.g., legally adult college students) may actually be deemed vulnerable because of undue coercion for testing by their parents or the threat of withholding financial support by their parents based on a testing decision inconsistent with the parent’s wishes. Alteration of the genetic counseling and testing process may be necessary depending on the situation, such as counseling and testing in terminally ill individuals who opt for testing for the benefit of their children, but given their impending death, results may have no impact on their own health care or may not be available before their death. In summary, genetic counseling and testing requires that the health care provider assess all individuals for any evidence of vulnerability, and if present, be sensitive to those issues, modify genetic counseling based on the specific circumstances, and avoid causing additional harm.

### Cascade Genetic Testing of Family Members

In cascade genetic testing, biological family members at risk of inheriting a familial pathogenic variant (previously identified in a relative) are offered genetic testing. The process is repeated, as additional pathogenic variant carriers are identified within a family. Cascade testing helps identify pathogenic variant carriers before cancer presentation, which allows for cancer prevention, early detection, risk reduction, and improved health outcomes.[104] Cascade testing protocols vary internationally. This section focuses on cascade testing in the United States.

#### Uptake of cascade genetic testing

The dissemination of genetic risk information, from the proband to at-risk relatives, is essential for the uptake of cascade testing. Traditionally, this has included discussions (between the genetics provider and the proband) about the importance of relaying results to at-risk relatives in the proband’s pedigree. Providers can supply the proband with a letter or educational materials to facilitate disclosure of genetic test results to family members.[105,106]

Most studies on the uptake of cascade testing were conducted in either hereditary breast and ovarian cancer (HBOC) or Lynch syndrome families. A systematic evidence review found that in HBOC families, the proband notified family members about the familial pathogenic variant 21% to 44% of the time. First-degree relatives (FDRs), females, and close family members were more likely to be informed about the familial variant. Follow-up testing rates varied depending on the study, with 15% to 57% undergoing cascade genetic testing overall.[107] In Lynch syndrome families, the proband notified family members about the familial pathogenic variant more often (range, 41% to 94%). One study reported that 70% of FDRs underwent cascade genetic testing.[107] However, a study from a gynecologic oncology clinic found that carriers had high rates of familial variant disclosure (87% of FDRs). This study also found that Lynch syndrome families had a lower cascade genetic testing rate than HBOC families (33% vs. 49%, respectively; P = .02).[108]

##### Barriers to cascade genetic testing

###### Communication barriers

Emotional barriers can influence the communication of pathogenic variant results to family members. These barriers can include the loss of a family member's contact information, the lack of a close emotional relationship with family members,[109] transmission of guilt,[110] anxiety about cancer risks in relatives,[110] concerns that family members would have difficulty understanding the results,[111] fears that relatives may have emotional distress after receiving results,[109] and negative impacts on family relationships/dynamics.[112-117] Similarly, one study found that patients who reported comfort with discussing health information (P = .012) and/or high communication strength within the family (P = .05) were more likely to disclose positive HBOC and Lynch syndrome genetic test results.[108] In a qualitative study that focused on family communication, ethnically diverse BRCA1/BRCA2 carriers received genetic counseling and testing through a county hospital or a tertiary cancer center. The center in which testing was performed had no influence on overall rates of genetic test result disclosure to family members (73%). However, individuals of African American heritage and individuals of Asian American/Pacific Islander heritage were less likely to disclose results to family members (47% and 70%, respectively) than White individuals (91%). African American individuals were also less likely to undergo genetic testing (odds ratio, 0.16; 95% confidence interval, 0.06–0.40).[118]

###### Information interpretation

In a retrospective study on FDRs of probands with pathogenic/likely pathogenic variants, 14% of FDRs who were given information about the proband's genetic test results found the information hard to understand. FDR recall of genetic test results was concordant with the actual test result in 82% of cases. However, 10% were unable to recall the test result.[119]

#### Strategies to facilitate cascade genetic testing

Several strategies have been proposed to facilitate genetic test results disclosure and cascade testing uptake in family members. These strategies have been studied and are discussed in the following sections.

##### Written material

The Finland Lynch Syndrome Registry studied communicating with at-risk family members through letters. Family members (N = 446) from 36 families who had a 50% chance of having Lynch syndrome were notified about this risk via letters, which offered genetic counseling and testing for the familial variant. Of the 446 family members, 347 underwent genetic counseling, with 75% of the entire cohort (n = 334) opting for genetic testing.[120]

##### Group counseling

Establishment of the Family Information Service at Creighton University provided group counseling sessions to at-risk relatives during educational sessions. Group sizes ranged from 15 to 75 individuals. Sessions were conducted by genetic nurses and counselors at locations that were convenient for enrolled family members. While the genetic testing uptake rate was not reported, these sessions considerably reduced one-on-one health care provider time, thus increasing the capacity of the genetics clinic.[121]

##### Proband training

Some groups studied strategies that prepared probands to disseminate genetic test results to at-risk relatives. A randomized, controlled trial trained participants using a six-step communication strategy. This approach involved identifying at-risk relatives, selecting a communication method, assessing family member knowledge, sharing the genetic test result, responding to family member reactions, and providing genetic counseling resources. There were no significant differences in the genetic test result dissemination rates between intervention (n = 137) and control groups (n = 112).[122]

A Dutch research group explored using a two-phased telephone motivational-interview intervention conducted by five trained psychosocial workers. Consultands (n = 144) had at least one relative eligible for cascade genetic testing or cancer screening. Phase 1 determined the agenda, confirmed which family members needed to be informed by the consultand, and explored current/planned result-sharing options. Phase 2 focused on sharing certain information, building motivation and self-efficacy in the consultand, and brainstorming ways to overcome dissemination barriers. Consultands found this strategy to be feasible and acceptable. A randomized study will evaluate whether this intervention increases genetic test result dissemination.[123]

An Australian randomized controlled trial evaluated the impact of telephone genetic counseling in individuals who were diagnosed with genetic conditions, individuals who had children with genetic conditions, or individuals who were pathogenic variant carriers. Telephone counseling occurred 2 to 3 times (over 12 months) in the intervention group (n = 45). These individuals were compared with those in the control group (n = 50). There were no significant differences in the number of relatives seeking genetic services.[124]

##### Low- or no-cost genetic testing

One study explored free genetic testing for at-risk relatives. In a cohort of BRCA1/BRCA2 carriers (n = 115) who had relatives eligible for free family member testing, 77% of participants disclosed results to all at-risk family members. Only 60% of FDRs and 47% of more-distant relatives underwent genetic testing.[125]

Genetic testing laboratories are exploring ways to reduce genetic testing barriers for family members, given the low cascade testing uptake rate.[107,108] Some laboratories offer low-cost (self-pay) genetic testing or no-cost genetic testing to FDRs within a specified time period (e.g., 90 or more days) after a pathogenic/likely pathogenic variant is reported in a family member.[126,127] Outcomes from these studies have not yet been reported.

One study performed hereditary cancer genetic testing based on solid tumor diagnoses. Testing was conducted in patients unselected for family history or national guideline–specified genetic testing. The proband's biological family members were offered no-cost genetic testing for 3 months after results were reported. At least one family member underwent genetic testing in 17.6% of eligible families. A median of two individuals per family were tested (range, 1–14 individuals), although the total number of family members eligible for testing was not reported.[128]

##### Online direct-to-consumer (DTC) testing

One DTC testing laboratory that performs a 30-gene cancer genetics panel offered reduced-cost ($50) testing to FDRs of individuals who tested positive for a pathogenic variant. Probands were emailed information about the family testing program. Those interested (n = 1,101) identified at-risk FDRs and provided their contact information. The laboratory sent emails to FDRs, inviting them to test using the same 30-gene panel (which included the pathogenic variants found in their relatives). After 1 year of follow-up, 48% of FDRs underwent genetic testing. Only 12% of FDRs who tested positive continued cascade testing of their own FDRs. Notably, 5% of FDRs had pathogenic variants in genes that differed from those found in their family members. Additionally, 16.8% of FDRs had a VUS.[129]

##### Direct provider-to-family testing

A systematic evidence review studied how genetic test results were reported to family members, using contact information provided by probands. Results showed that the number of probands tested was greater than the number of relatives who were notified about results. Four additional studies reported that relatives did not understand genetic test results. However, when these individuals were sufficiently informed by health care providers, most opted to test.[107]

Similarly, in a study of 30 probands with a pathogenic variant, 114 at-risk relatives were identified. Ultimately, probands gave permission for the study coordinators to contact 102 at-risk relatives. Ninety-three percent (95 of 102) of those relatives were successfully contacted by a member of the genetics team, 97% (92) agreed to genetic counseling, 86% (82) agreed to genetic testing, and 70% (66) tested for the familial pathogenic variant.[104]

When genetic testing is conducted in a clinical setting, there may be additional aspects to consider before contacting family members, like billing and institutional privacy regulations.

##### Chatbots

Chatbots use artificial intelligence to create an online avatar that can speak to users, simulating real conversations based on pre-established text-based dialogues.[130] Chatbots are being explored as a tool that could help answer questions from family members about cascade testing.

These studies reported limitations in cascade testing uptake and genetic test results dissemination when probands notified family members about genetic test results. An optimal results-sharing strategy has not been reported.[131]

#### Ethical, legal, and social issues

Ethical, legal, and social issues related to cascade genetic testing, like duty to warn and results disclosure to at-risk relatives, are discussed in the Ethical, Legal, and Social Implications section.

### References

Robson ME, Storm CD, Weitzel J, et al.: American Society of Clinical Oncology policy statement update: genetic and genomic testing for cancer susceptibility. J Clin Oncol 28 (5): 893-901, 2010.20065170
Robson ME, Bradbury AR, Arun B, et al.: American Society of Clinical Oncology Policy Statement Update: Genetic and Genomic Testing for Cancer Susceptibility. J Clin Oncol 33 (31): 3660-7, 2015.26324357
Gustafson SL, Raymond VM, Marvin ML, et al.: Outcomes of genetic evaluation for hereditary cancer syndromes in unaffected individuals. Fam Cancer 14 (1): 167-74, 2015.25245322
Berliner JL, Cummings SA, Boldt Burnett B, et al.: Risk assessment and genetic counseling for hereditary breast and ovarian cancer syndromes-Practice resource of the National Society of Genetic Counselors. J Genet Couns 30 (2): 342-360, 2021.33410258
Clain E, Trosman JR, Douglas MP, et al.: Availability and payer coverage of BRCA1/2 tests and gene panels. Nat Biotechnol 33 (9): 900-2, 2015.26348951
Walcott FL, Dunn BK: Legislation in the genomic era: the Affordable Care Act and genetic testing for cancer risk assessment. Genet Med 17 (12): 962-4, 2015.25741860
The Center for Consumer Information & Insurance Oversight: Affordable Care Act Implementation FAQs - Set 12. Baltimore, Md: Centers for Medicare & Medicaid Services, 2013. Available online (https://www.cms.gov/CCIIO/Resources/Fact-Sheets-and-FAQs/aca_implementation_faqs12.html). Last accessed December 9, 2024.
Facing Our Risk of Cancer Empowered (FORCE): Paying for Genetic Services. Tampa, FL: FORCE, 2016. Available online (http://www.facingourrisk.org/understanding-brca-and-hboc/information/finding-health-care/paying_for_testing/basics/medicare_and_genetic_testing.php#text). Last accessed December 9, 2024.
Offit K, Kohut K, Clagett B, et al.: Cancer genetic testing and assisted reproduction. J Clin Oncol 24 (29): 4775-82, 2006.16840542
Offit K, Sagi M, Hurley K: Preimplantation genetic diagnosis for cancer syndromes: a new challenge for preventive medicine. JAMA 296 (22): 2727-30, 2006.17164459
Wang CW, Hui EC: Ethical, legal and social implications of prenatal and preimplantation genetic testing for cancer susceptibility. Reprod Biomed Online 19 (Suppl 2): 23-33, 2009.19891845
Meyer S, Tischkowitz M, Chandler K, et al.: Fanconi anaemia, BRCA2 mutations and childhood cancer: a developmental perspective from clinical and epidemiological observations with implications for genetic counselling. J Med Genet 51 (2): 71-5, 2014.24259538
Sawyer SL, Tian L, Kähkönen M, et al.: Biallelic mutations in BRCA1 cause a new Fanconi anemia subtype. Cancer Discov 5 (2): 135-42, 2015.25472942
Rich TA, Liu M, Etzel CJ, et al.: Comparison of attitudes regarding preimplantation genetic diagnosis among patients with hereditary cancer syndromes. Fam Cancer 13 (2): 291-9, 2014.24072553
Frank TS, Deffenbaugh AM, Reid JE, et al.: Clinical characteristics of individuals with germline mutations in BRCA1 and BRCA2: analysis of 10,000 individuals. J Clin Oncol 20 (6): 1480-90, 2002.11896095 21893312
Nieuwenhuis MH, Vasen HF: Correlations between mutation site in APC and phenotype of familial adenomatous polyposis (FAP): a review of the literature. Crit Rev Oncol Hematol 61 (2): 153-61, 2007.17064931
Knudsen AL, Bülow S, Tomlinson I, et al.: Attenuated familial adenomatous polyposis: results from an international collaborative study. Colorectal Dis 12 (10 Online): e243-9, 2010.20105204
Offit K, Bradbury A, Storm C, et al.: Gene patents and personalized cancer care: impact of the Myriad case on clinical oncology. J Clin Oncol 31 (21): 2743-8, 2013.23766521
Robson M: Multigene panel testing: planning the next generation of research studies in clinical cancer genetics. J Clin Oncol 32 (19): 1987-9, 2014.24868020
Domchek SM, Bradbury A, Garber JE, et al.: Multiplex genetic testing for cancer susceptibility: out on the high wire without a net? J Clin Oncol 31 (10): 1267-70, 2013.23460708
Hiraki S, Rinella ES, Schnabel F, et al.: Cancer risk assessment using genetic panel testing: considerations for clinical application. J Genet Couns 23 (4): 604-17, 2014.24599651
Cragun D, Radford C, Dolinsky JS, et al.: Panel-based testing for inherited colorectal cancer: a descriptive study of clinical testing performed by a US laboratory. Clin Genet 86 (6): 510-20, 2014.24506336
Couch FJ, Hart SN, Sharma P, et al.: Inherited mutations in 17 breast cancer susceptibility genes among a large triple-negative breast cancer cohort unselected for family history of breast cancer. J Clin Oncol 33 (4): 304-11, 2015.25452441
LaDuca H, Stuenkel AJ, Dolinsky JS, et al.: Utilization of multigene panels in hereditary cancer predisposition testing: analysis of more than 2,000 patients. Genet Med 16 (11): 830-7, 2014.24763289
Kurian AW, Hare EE, Mills MA, et al.: Clinical evaluation of a multiple-gene sequencing panel for hereditary cancer risk assessment. J Clin Oncol 32 (19): 2001-9, 2014.24733792
Tung N, Battelli C, Allen B, et al.: Frequency of mutations in individuals with breast cancer referred for BRCA1 and BRCA2 testing using next-generation sequencing with a 25-gene panel. Cancer 121 (1): 25-33, 2015.25186627
Moran O, Nikitina D, Royer R, et al.: Revisiting breast cancer patients who previously tested negative for BRCA mutations using a 12-gene panel. Breast Cancer Res Treat 161 (1): 135-142, 2017.27798748
Frey MK, Kim SH, Bassett RY, et al.: Rescreening for genetic mutations using multi-gene panel testing in patients who previously underwent non-informative genetic screening. Gynecol Oncol 139 (2): 211-5, 2015.26296696
Lincoln SE, Kobayashi Y, Anderson MJ, et al.: A Systematic Comparison of Traditional and Multigene Panel Testing for Hereditary Breast and Ovarian Cancer Genes in More Than 1000 Patients. J Mol Diagn 17 (5): 533-44, 2015.26207792
Desmond A, Kurian AW, Gabree M, et al.: Clinical Actionability of Multigene Panel Testing for Hereditary Breast and Ovarian Cancer Risk Assessment. JAMA Oncol 1 (7): 943-51, 2015.26270727
Kapoor NS, Curcio LD, Blakemore CA, et al.: Multigene Panel Testing Detects Equal Rates of Pathogenic BRCA1/2 Mutations and has a Higher Diagnostic Yield Compared to Limited BRCA1/2 Analysis Alone in Patients at Risk for Hereditary Breast Cancer. Ann Surg Oncol 22 (10): 3282-8, 2015.26219241
Ricker C, Culver JO, Lowstuter K, et al.: Increased yield of actionable mutations using multi-gene panels to assess hereditary cancer susceptibility in an ethnically diverse clinical cohort. Cancer Genet 209 (4): 130-7, 2016.26908360
Hermel DJ, McKinnon WC, Wood ME, et al.: Multi-gene panel testing for hereditary cancer susceptibility in a rural Familial Cancer Program. Fam Cancer 16 (1): 159-166, 2017.27401692
Eliade M, Skrzypski J, Baurand A, et al.: The transfer of multigene panel testing for hereditary breast and ovarian cancer to healthcare: What are the implications for the management of patients and families? Oncotarget 8 (2): 1957-1971, 2017.27779110
Yurgelun MB, Allen B, Kaldate RR, et al.: Identification of a Variety of Mutations in Cancer Predisposition Genes in Patients With Suspected Lynch Syndrome. Gastroenterology 149 (3): 604-13.e20, 2015.25980754
Susswein LR, Marshall ML, Nusbaum R, et al.: Pathogenic and likely pathogenic variant prevalence among the first 10,000 patients referred for next-generation cancer panel testing. Genet Med 18 (8): 823-32, 2016.26681312
Shirts BH, Casadei S, Jacobson AL, et al.: Improving performance of multigene panels for genomic analysis of cancer predisposition. Genet Med 18 (10): 974-81, 2016.26845104
Caswell-Jin JL, Gupta T, Hall E, et al.: Racial/ethnic differences in multiple-gene sequencing results for hereditary cancer risk. Genet Med 20 (2): 234-239, 2018.28749474
Rosenthal ET, Bernhisel R, Brown K, et al.: Clinical testing with a panel of 25 genes associated with increased cancer risk results in a significant increase in clinically significant findings across a broad range of cancer histories. Cancer Genet 218-219: 58-68, 2017.29153097
Roberts ME, Susswein LR, Janice Cheng W, et al.: Ancestry-specific hereditary cancer panel yields: Moving toward more personalized risk assessment. J Genet Couns 29 (4): 598-606, 2020.32227564
Fecteau H, Vogel KJ, Hanson K, et al.: The evolution of cancer risk assessment in the era of next generation sequencing. J Genet Couns 23 (4): 633-9, 2014.24756768
Hall MJ, Forman AD, Pilarski R, et al.: Gene panel testing for inherited cancer risk. J Natl Compr Canc Netw 12 (9): 1339-46, 2014.25190699
Easton DF, Pharoah PD, Antoniou AC, et al.: Gene-panel sequencing and the prediction of breast-cancer risk. N Engl J Med 372 (23): 2243-57, 2015.26014596
Eggington JM, Bowles KR, Moyes K, et al.: A comprehensive laboratory-based program for classification of variants of uncertain significance in hereditary cancer genes. Clin Genet 86 (3): 229-37, 2014.24304220
Wolfe Schneider K, Anguiano A, Axell L, et al.: Collaboration of colorado cancer genetic counselors to integrate next generation sequencing panels into clinical practice. J Genet Couns 23 (4): 640-6, 2014.24781714
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 2.2024. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed September 18, 2024.
Tung N, Domchek SM, Stadler Z, et al.: Counselling framework for moderate-penetrance cancer-susceptibility mutations. Nat Rev Clin Oncol 13 (9): 581-8, 2016.27296296
Hudson KL, Murphy JA, Kaufman DJ, et al.: Oversight of US genetic testing laboratories. Nat Biotechnol 24 (9): 1083-90, 2006.16964214
Schwartz MK: Genetic testing and the clinical laboratory improvement amendments of 1988: present and future. Clin Chem 45 (5): 739-45, 1999.10222376
Javitt GH, Hudson K: Federal neglect: regulation of genetic testing. Issues Sci Technol 22: 58-66, 2006. Also available online (http://www.issues.org/22-3/javitt/). Last accessed December 9, 2024.
McGovern MM, Benach M, Wallenstein S, et al.: Personnel standards and quality assurance practices of biochemical genetic testing laboratories in the United States. Arch Pathol Lab Med 127 (1): 71-6, 2003.12521371
McGovern MM, Elles R, Beretta I, et al.: Report of an international survey of molecular genetic testing laboratories. Community Genet 10 (3): 123-31, 2007.17575456
Ferreira-Gonzalez A, Teutsch S, Williams MS, et al.: US system of oversight for genetic testing: a report from the Secretary's Advisory Committee on Genetics, Health and Society. Per Med 5 (5): 521-528, 2008.20490368
Food and Drug Administration: Notification to Congress: FDA’s Laboratory Developed Tests Framework. Silver Spring, Md: Food and Drug Administration, 2014. Available online (https://www.fda.gov/media/89316/download). Last accessed December 9, 2024.
U.S. Food and Drug Administration: FDA allows marketing of first direct-to-consumer tests that provide genetic risk information for certain conditions. Silver Spring, Md: U.S. Food and Drug Administration, 2017. Available online (https://www.fda.gov/NewsEvents/Newsroom/PressAnnouncements/ucm551185.htm). Last accessed December 9, 2024.
Wanner M: Genomes Versus Exomes Versus Genotypes. Bar Harbor, Me: The Jackson Library, 2016. Available online (https://www.jax.org/news-and-insights/jax-blog/2016/september/genomes-versus-exomes-versus-genotypes#). Last accessed December 9, 2024.
U.S. Food and Drug Administration: FDA News Release: FDA Roundup (September 1, 2023). 2023. Available online (https://www.fda.gov/news-events/press-announcements/fda-roundup-september-1-2023). Last accessed December 9, 2024.
U.S. Food and Drug Administration: FDA authorizes, with special controls, direct-to-consumer test that reports three mutations in the BRCA breast cancer genes. Silver Spring, Md: U.S. Food and Drug Administration, 2018. Available online (https://www.fda.gov/NewsEvents/Newsroom/PressAnnouncements/ucm599560.htm). Last accessed December 9, 2024.
Desai NV, Barrows ED, Nielsen SM, et al.: Retrospective Cohort Study on the Limitations of Direct-to-Consumer Genetic Screening in Hereditary Breast and Ovarian Cancer. JCO Precis Oncol 7: e2200695, 2023.37535880
Ramos E, Weissman SM: The dawn of consumer-directed testing. Am J Med Genet C Semin Med Genet 178 (1): 89-97, 2018.29512889
Kilbride MK, Bradbury AR: Evaluating Web-Based Direct-to-Consumer Genetic Tests for Cancer Susceptibility. JCO Precis Oncol 4: , 2020.34970636
Couch FJ, Nathanson KL, Offit K: Two decades after BRCA: setting paradigms in personalized cancer care and prevention. Science 343 (6178): 1466-70, 2014.24675953
Bellcross CA, Page PZ, Meaney-Delman D: Direct-to-consumer personal genome testing and cancer risk prediction. Cancer J 18 (4): 293-302, 2012 Jul-Aug.22846729
Swan M: Multigenic condition risk assessment in direct-to-consumer genomic services. Genet Med 12 (5): 279-88, 2010.20474084
Kalf RR, Mihaescu R, Kundu S, et al.: Variations in predicted risks in personal genome testing for common complex diseases. Genet Med 16 (1): 85-91, 2014.23807614
Aiyar L, Shuman C, Hayeems R, et al.: Risk estimates for complex disorders: comparing personal genome testing and family history. Genet Med 16 (3): 231-7, 2014.24009002
Heald B, Edelman E, Eng C: Prospective comparison of family medical history with personal genome screening for risk assessment of common cancers. Eur J Hum Genet 20 (5): 547-51, 2012.22215421
Bloss CS, Topol EJ, Schork NJ: Association of direct-to-consumer genome-wide disease risk estimates and self-reported disease. Genet Epidemiol 36 (1): 66-70, 2012.22127769
Gail MH, Brinton LA, Byar DP, et al.: Projecting individualized probabilities of developing breast cancer for white females who are being examined annually. J Natl Cancer Inst 81 (24): 1879-86, 1989.2593165 90079979
McCarthy AM, Armstrong K, Handorf E, et al.: Incremental impact of breast cancer SNP panel on risk classification in a screening population of white and African American women. Breast Cancer Res Treat 138 (3): 889-98, 2013.23474973
Mealiffe ME, Stokowski RP, Rhees BK, et al.: Assessment of clinical validity of a breast cancer risk model combining genetic and clinical information. J Natl Cancer Inst 102 (21): 1618-27, 2010.20956782
Glusman G, Cariaso M, Jimenez R, et al.: Low budget analysis of Direct-To-Consumer genomic testing familial data. F1000Res 1: 3, 2012.24627758
Cariaso M, Lennon G: SNPedia: a wiki supporting personal genome annotation, interpretation and analysis. Nucleic Acids Res 40 (Database issue): D1308-12, 2012.22140107
Tandy-Connor S, Guiltinan J, Krempely K, et al.: False-positive results released by direct-to-consumer genetic tests highlight the importance of clinical confirmation testing for appropriate patient care. Genet Med 20 (12): 1515-1521, 2018.29565420
Berg JS, Khoury MJ, Evans JP: Deploying whole genome sequencing in clinical practice and public health: meeting the challenge one bin at a time. Genet Med 13 (6): 499-504, 2011.21558861
Richards S, Aziz N, Bale S, et al.: Standards and guidelines for the interpretation of sequence variants: a joint consensus recommendation of the American College of Medical Genetics and Genomics and the Association for Molecular Pathology. Genet Med 17 (5): 405-24, 2015.25741868
McCabe LL, McCabe ER: Direct-to-consumer genetic testing: access and marketing. Genet Med 6 (1): 58-9, 2004 Jan-Feb.14726811
Bansback N, Sizto S, Guh D, et al.: The effect of direct-to-consumer genetic tests on anticipated affect and health-seeking behaviors: a pilot survey. Genet Test Mol Biomarkers 16 (10): 1165-71, 2012.22931244
Kaufman DJ, Bollinger JM, Dvoskin RL, et al.: Risky business: risk perception and the use of medical services among customers of DTC personal genetic testing. J Genet Couns 21 (3): 413-22, 2012.22278220
Bloss CS, Schork NJ, Topol EJ: Effect of direct-to-consumer genomewide profiling to assess disease risk. N Engl J Med 364 (6): 524-34, 2011.21226570
van der Wouden CH, Carere DA, Maitland-van der Zee AH, et al.: Consumer Perceptions of Interactions With Primary Care Providers After Direct-to-Consumer Personal Genomic Testing. Ann Intern Med 164 (8): 513-22, 2016.26928821
Carere DA, VanderWeele T, Moreno TA, et al.: The impact of direct-to-consumer personal genomic testing on perceived risk of breast, prostate, colorectal, and lung cancer: findings from the PGen study. BMC Med Genomics 8: 63, 2015.26468061
Gray SW, Gollust SE, Carere DA, et al.: Personal Genomic Testing for Cancer Risk: Results From the Impact of Personal Genomics Study. J Clin Oncol 35 (6): 636-644, 2017.27937091
ACMG Board of Directors: Direct-to-consumer genetic testing: a revised position statement of the American College of Medical Genetics and Genomics. Genet Med 18 (2): 207-8, 2016.26681314
Jiang S, Liberti L, Lebo D: Direct-to-Consumer Genetic Testing: A Comprehensive Review. Ther Innov Regul Sci 57 (6): 1190-1198, 2023.37589855
Geller G, Botkin JR, Green MJ, et al.: Genetic testing for susceptibility to adult-onset cancer. The process and content of informed consent. JAMA 277 (18): 1467-74, 1997.9145720 97291106
Hudson KL, Holohan MK, Collins FS: Keeping pace with the times--the Genetic Information Nondiscrimination Act of 2008. N Engl J Med 358 (25): 2661-3, 2008.18565857
Geller G, Doksum T, Bernhardt BA, et al.: Participation in breast cancer susceptibility testing protocols: influence of recruitment source, altruism, and family involvement on women's decisions. Cancer Epidemiol Biomarkers Prev 8 (4 Pt 2): 377-83, 1999.10207643 99224050
American College of Medical Genetics: Genetic susceptibility to breast and ovarian cancer: assessment, counseling and testing guidelines. New York State Department of Health, American College of Medical Genetics Foundation, 1999.
McKinnon WC, Baty BJ, Bennett RL, et al.: Predisposition genetic testing for late-onset disorders in adults. A position paper of the National Society of Genetic Counselors. JAMA 278 (15): 1217-20, 1997.9333247 97472422
Phillips A, Niemiec E, Howard HC, et al.: Communicating genetic information to family members: analysis of consent forms for diagnostic genomic sequencing. Eur J Hum Genet 28 (9): 1160-1167, 2020.32341470
Bradbury AR, Patrick-Miller L, Egleston B, et al.: Parent opinions regarding the genetic testing of minors for BRCA1/2. J Clin Oncol 28 (21): 3498-505, 2010.20567018
O'Neill SC, Peshkin BN, Luta G, et al.: Primary care providers' willingness to recommend BRCA1/2 testing to adolescents. Fam Cancer 9 (1): 43-50, 2010.19390990
Nelson RM, Botkjin JR, Kodish ED, et al.: Ethical issues with genetic testing in pediatrics. Pediatrics 107 (6): 1451-5, 2001.11389275
Points to consider: ethical, legal, and psychosocial implications of genetic testing in children and adolescents. American Society of Human Genetics Board of Directors, American College of Medical Genetics Board of Directors. Am J Hum Genet 57 (5): 1233-41, 1995.7485175 96026119
Wertz DC, Fanos JH, Reilly PR: Genetic testing for children and adolescents. Who decides? JAMA 272 (11): 875-81, 1994.8078166 94358987
Field M, Shanley S, Kirk J: Inherited cancer susceptibility syndromes in paediatric practice. J Paediatr Child Health 43 (4): 219-29, 2007.17444822
Tischkowitz M, Rosser E: Inherited cancer in children: practical/ethical problems and challenges. Eur J Cancer 40 (16): 2459-70, 2004.15519520
Fanos JH: Developmental tasks of childhood and adolescence: implications for genetic testing. Am J Med Genet 71 (1): 22-8, 1997.9215763
Bernhardt BA, Tambor ES, Fraser G, et al.: Parents' and children's attitudes toward the enrollment of minors in genetic susceptibility research: implications for informed consent. Am J Med Genet A 116 (4): 315-23, 2003.12522783
European Society of Human Genetics: Genetic testing in asymptomatic minors: Recommendations of the European Society of Human Genetics. Eur J Hum Genet 17 (6): 720-1, 2009.19277059
Borry P, Evers-Kiebooms G, Cornel MC, et al.: Genetic testing in asymptomatic minors: background considerations towards ESHG Recommendations. Eur J Hum Genet 17 (6): 711-9, 2009.19277061
Resta R, Biesecker BB, Bennett RL, et al.: A new definition of Genetic Counseling: National Society of Genetic Counselors' Task Force report. J Genet Couns 15 (2): 77-83, 2006.16761103
Frey MK, Kahn RM, Chapman-Davis E, et al.: Prospective Feasibility Trial of a Novel Strategy of Facilitated Cascade Genetic Testing Using Telephone Counseling. J Clin Oncol 38 (13): 1389-1397, 2020.31922918
Dheensa S, Fenwick A, Shkedi-Rafid S, et al.: Health-care professionals' responsibility to patients' relatives in genetic medicine: a systematic review and synthesis of empirical research. Genet Med 18 (4): 290-301, 2016.26110233
Weaver M: The Double Helix: Applying an Ethic of Care to the Duty to Warn Genetic Relatives of Genetic Information. Bioethics 30 (3): 181-7, 2016.26194147
Menko FH, Ter Stege JA, van der Kolk LE, et al.: The uptake of presymptomatic genetic testing in hereditary breast-ovarian cancer and Lynch syndrome: a systematic review of the literature and implications for clinical practice. Fam Cancer 18 (1): 127-135, 2019.29846880
Griffin NE, Buchanan TR, Smith SH, et al.: Low rates of cascade genetic testing among families with hereditary gynecologic cancer: An opportunity to improve cancer prevention. Gynecol Oncol 156 (1): 140-146, 2020.31780235
Landsbergen K, Verhaak C, Kraaimaat F, et al.: Genetic uptake in BRCA-mutation families is related to emotional and behavioral communication characteristics of index patients. Fam Cancer 4 (2): 115-9, 2005.15951961
Lerman C, Croyle RT, Tercyak KP, et al.: Genetic testing: psychological aspects and implications. J Consult Clin Psychol 70 (3): 784-97, 2002.12090383
Stoffel EM, Ford B, Mercado RC, et al.: Sharing genetic test results in Lynch syndrome: communication with close and distant relatives. Clin Gastroenterol Hepatol 6 (3): 333-8, 2008.18258490
Claes E, Evers-Kiebooms G, Boogaerts A, et al.: Communication with close and distant relatives in the context of genetic testing for hereditary breast and ovarian cancer in cancer patients. Am J Med Genet 116A (1): 11-9, 2003.12476445 22363138
Hughes C, Lerman C, Schwartz M, et al.: All in the family: evaluation of the process and content of sisters' communication about BRCA1 and BRCA2 genetic test results. Am J Med Genet 107 (2): 143-50, 2002.11807889 21665543
Kenen R, Arden-Jones A, Eeles R: We are talking, but are they listening? Communication patterns in families with a history of breast/ovarian cancer (HBOC). Psychooncology 13 (5): 335-45, 2004.15133774
MacDonald DJ: Genetic predisposition testing for cancer: effects on families' lives. Holist Nurs Pract 12 (3): 9-19, 1998.9624953
McGivern B, Everett J, Yager GG, et al.: Family communication about positive BRCA1 and BRCA2 genetic test results. Genet Med 6 (6): 503-9, 2004 Nov-Dec.15545746
Sermijn E, Goelen G, Teugels E, et al.: The impact of proband mediated information dissemination in families with a BRCA1/2 gene mutation. J Med Genet 41 (3): e23, 2004.14985394
Fehniger J, Lin F, Beattie MS, et al.: Family communication of BRCA1/2 results and family uptake of BRCA1/2 testing in a diverse population of BRCA1/2 carriers. J Genet Couns 22 (5): 603-12, 2013.23666114
Daly MB, Montgomery S, Bingler R, et al.: Communicating genetic test results within the family: Is it lost in translation? A survey of relatives in the randomized six-step study. Fam Cancer 15 (4): 697-706, 2016.26897130
Aktan-Collan K, Mecklin JP, Järvinen H, et al.: Predictive genetic testing for hereditary non-polyposis colorectal cancer: uptake and long-term satisfaction. Int J Cancer 89 (1): 44-50, 2000.10719730 20182649
Lynch HT: Family information service and hereditary cancer. Cancer 91 (4): 625-8, 2001.11241226
Montgomery SV, Barsevick AM, Egleston BL, et al.: Preparing individuals to communicate genetic test results to their relatives: report of a randomized control trial. Fam Cancer 12 (3): 537-46, 2013.23420550
de Geus E, Eijzenga W, Menko FH, et al.: Design and Feasibility of an Intervention to Support Cancer Genetic Counselees in Informing their At-Risk Relatives. J Genet Couns 25 (6): 1179-1187, 2016.27103421
Hodgson J, Metcalfe S, Gaff C, et al.: Outcomes of a randomised controlled trial of a complex genetic counselling intervention to improve family communication. Eur J Hum Genet 24 (3): 356-60, 2016.26130486
Finlay E, Stopfer JE, Burlingame E, et al.: Factors determining dissemination of results and uptake of genetic testing in families with known BRCA1/2 mutations. Genet Test 12 (1): 81-91, 2008.18373407
Invitae: Family follow-up testing. 2020. Available online. (https://www.invitae.com/en/family/) Last accessed December 9, 2024.
Color Health, Inc: Color's Family Testing Program. 2021. Available online (https://www.color.com/learn/family-genetic-testing-program). Last accessed December 9, 2024.
Samadder NJ, Riegert-Johnson D, Boardman L, et al.: Comparison of Universal Genetic Testing vs Guideline-Directed Targeted Testing for Patients With Hereditary Cancer Syndrome. JAMA Oncol 7 (2): 230-237, 2021.33126242
Caswell-Jin JL, Zimmer AD, Stedden W, et al.: Cascade Genetic Testing of Relatives for Hereditary Cancer Risk: Results of an Online Initiative. J Natl Cancer Inst 111 (1): 95-98, 2019.30239769
Gordon ES, Babu D, Laney DA: The future is now: Technology's impact on the practice of genetic counseling. Am J Med Genet C Semin Med Genet 178 (1): 15-23, 2018.29512937
Roberts MC, Dotson WD, DeVore CS, et al.: Delivery Of Cascade Screening For Hereditary Conditions: A Scoping Review Of The Literature. Health Aff (Millwood) 37 (5): 801-808, 2018.29733730

## Risk Communication

Specific clinical programs for risk management may be offered to individuals with an increased genetic risk of cancer. These programs may differ from those offered to individuals of average risk in several ways: screening may be initiated at an earlier age or involve shorter screening intervals; screening strategies not in routine use, such as screening for ovarian cancer, may be offered; and interventions to reduce cancer risk, such as risk-reducing surgery, may be offered. Current recommendations are summarized in the PDQ summaries addressing the genetics of specific cancers.

The goal of genetic education and counseling is to help individuals understand their personal risk status, recognize their options for cancer risk management, and explore their feelings regarding their personal risk status. Counseling focuses on obtaining and giving information, promoting autonomous decision making, and facilitating informed consent if genetic testing is pursued.

Optimally, education and counseling about cancer risk includes providing the following information:

- Purpose, strengths, and limitations of cancer risk assessment.
- Basic genetics and patterns of inheritance.
- Genetic basis of cancer.
- Clinical features of relevant hereditary cancer syndromes.
- Evidence of a hereditary cancer syndrome from the consultand's personal and family history.
- Options for clarifying cancer risk, including genetic testing, if indicated.
- Options available for risk management, including data (or lack of data) on the efficacy of different measures for early detection and risk reduction.
- Signs and symptoms of cancer.

When a clinically valid genetic test is available, education and counseling for genetic testing typically includes the following:

- Risk of having a pathogenic variant and patterns of transmission.
- Alternatives to genetic testing.
- Risks, benefits, and limitations of genetic testing, including psychological and discriminatory risks.
- Possible test outcomes, including likelihood of uninformative results and identifying variants of uncertain significance.
- Sensitivity of the genetic test, including the techniques utilized to perform the test and their associated limitations.
- Health care management options based on possible test results.
- Implications for children and other family members based on pattern of transmission.
- Dissemination of risk and genetic information to family members.
- Cost associated with testing, counseling, medical management, and options for insurance coverage.
- How genetic information and genetic test results will be recorded in the medical record.
- Specimen storage and reuse, if applicable.

If a second session is held to disclose and interpret genetic test results, education and counseling focuses on the following:

- Interpretation of test results.
- Discussion of further testing that may clarify risk (e.g., large rearrangement testing and testing the other genes based on the patient's differential cancer syndrome list).
- Assessment of the emotional and behavioral responses to genetic test results.
- Recommendations for coping and communication strategies to address issues related to cancer risk.
- Cancer risk management recommendations.
- Risk analysis and dissemination of risk results to family members.

The process of counseling may require more than one visit to address medical, genetic testing, and psychosocial support issues. Additional case-related preparation time is spent before and after the consultation sessions to obtain and review medical records, complete case documentation, seek information about differential diagnoses, identify appropriate laboratories for genetic tests, find patient support groups, research resources, and communicate with or refer to other specialists.[1]

Information about inherited risk of cancer is growing rapidly. Many of the issues discussed in a counseling session may need to be revisited as new information emerges. At the end of the counseling process, individuals are typically reminded of the possibility that future research may provide new options and/or new information on risk. Individuals may be advised to check in with the health care provider periodically to determine whether new information is sufficient to merit an additional counseling session. The obligation of health care providers to recontact individuals when new genetic testing or treatment options are available is controversial, and standards have not been established.[2,3]

### Methods of Risk Presentation

Using probability to communicate risk may overestimate risk certainty; this is especially true when risk estimates have wide confidence intervals or when the patient has characteristics that differ greatly from that of the sample that the risk estimate was based on. Finally, there are wide variations in individuals’ level of understanding of mathematical concepts (i.e., numeracy). For all the above reasons, conveying risk in multiple ways, both numerically and verbally, with discussion of important caveats, may be a useful strategy to increase risk comprehension. The numerical format that facilitates the best understanding is natural frequencies because frequencies include information concerning the denominator, the reference group to which the individual may refer. In general, logarithmic scales are to be avoided.[4] Additionally, important “contextual” risks may be included with the frequency in order to increase risk comprehension; these may include how the person’s risk compares with those who do not have the risk factor in question and the risks associated with common hazards, such as being in a car accident. Additional suggestions include being consistent in risk formats (do not mix odds and percentages), using the same denominator across risk estimates, avoiding decimal points, including base rate information, and providing more explanation if the risk is less than 1%.

The communication of risk may be numerical or visual. Use of multiple strategies may increase comprehension and retention of cancer genetic risk information.[4] Recently, use of visual risk communication strategies has increased (e.g., histograms, pie charts, and Venn diagrams). Visual depictions of risk may be very useful when working with visual learners, but research that confirms this is lacking.[5,6] A study published in 2008 examined the use of two different visual aids to communicate breast cancer risk. Women at an increased risk of breast cancer were randomized to receive feedback via a bar graph alone or a bar graph plus a frequency diagram (i.e., highlighted human figures). Overall results indicated that there were no differences in improved accuracy of risk perception between the two groups. However, there was a greater improvement in accuracy of risk perception among the group of women who inaccurately perceived very high risk at baseline and received both visual aids.[7]

### Communication Strategies

Studies have examined novel channels to communicate genetic cancer risk information, deliver psychosocial support, and standardize the genetic counseling process for individuals at increased risk of cancer.[8-15] Much of this literature has attempted to make the genetic counseling session more efficient or to limit the need for the counselor to address basic genetic principles in the session to free up time for the client’s personal and emotional concerns about his or her risk. For example, the receipt of genetic feedback for BRCA1/BRCA2 and mismatch repair gene testing by letter, rather than a face-to-face genetic counseling feedback session, has been investigated.[16] Other modalities include the development of patient assessments or checklists, CD-ROM programs, and interactive computer programs.

A prospective study evaluated the effects of a CD-ROM decisional support aid for microsatellite instability (MSI) tumor testing in 239 colorectal cancer patients who met the revised Bethesda criteria but who did not meet the Amsterdam criteria.[17] The study also tested a theoretical model of factors influencing decisional conflict surrounding decisions to pursue MSI tumor testing. Within the study, half of the sample was randomly assigned to receive a brief description of MSI testing within the clinical encounter, and the other half was provided the CD-ROM decisional support aid in addition to the brief description. The CD-ROM and brief description intervention increased knowledge about MSI testing more than the brief description alone did. As a result, participants felt more prepared to make a decision about the test and had increased perceived benefits of MSI testing.

Other innovative strategies include educational materials and interactive computer technology. In one study, a 13-page color communication aid using a diverse format for conveying risk, including graphic representations and verbal descriptions, was developed.[11] The authors evaluated the influence of the communication aid in 27 women who were at high risk of having a BRCA1/BRCA2 pathogenic variant. They compared these women with a sample of 107 women who received standard genetic counseling. Improvements in genetic knowledge and accuracy of risk perception were documented in those who had read the aid. There were no differences in anxiety or depression between groups. Personalized, interactive electronic materials have also been developed to aid in genetic education and counseling.[12,13] In one study, an interactive computer education program available prior to the genetic counseling session was compared with genetic counseling alone in women undergoing counseling for BRCA1/BRCA2 testing.[13] Use of the computer program prior to genetic counseling reduced face-time with the genetic counselor, particularly for those at lower risk of a BRCA1/BRCA2 pathogenic variant. Many of the counselors reported that their client’s use of the computer program allowed them to be more efficient and to reallocate time spent in the sessions to clients’ unique concerns.

Videoconferencing is an innovative strategy to facilitate genetic counseling sessions with clients who cannot travel to specialized clinic settings. In 37 individuals in the United Kingdom, real-time video conferencing was compared with face-to-face counseling sessions; both methods were found to improve knowledge and reduce anxiety levels.[14] Similarly, teleconferencing sessions, in which the client and genetic specialists talked with each other in real time, were used in rural Maine communities [15] for pediatric genetic consults. These sessions were used to convey genetic information and developmental delays. These sessions resulted in comparable decision-making confidence and session satisfaction when contrasted with in-person consultations. An Australian study compared the experiences of 106 women who received hereditary breast and ovarian cancer (HBOC) genetic counseling via videoconferencing with the experiences of 89 women who received counseling face to face. Pre- and 1-month postcounseling assessments revealed no significant differences in knowledge gains, satisfaction, cancer-specific anxiety, generalized anxiety, depression, and perceived empathy of the genetic counselor.[18]

### Posttest Education and Result Notification

Posttest counseling may include consideration of the implications of the test results for other family members. It has been suggested that some individuals affected by an inherited disorder agree to have genetic testing performed in order to acquire information that could be shared with family members. There is evidence that implementation of a follow-up counseling program with the proband, after test results are revealed, will significantly increase the proportion of relatives informed of their genetic risk. Follow-up counseling may include telephone conversations with the proband verifying which family members have been contacted and an offer to assist with conveying information to family members.[19] Some experts have suggested that if a test result is positive, plans should be made at this time for the notification, education, and counseling of other relatives based on the test result of the individual. Written materials, brochures, or personal letters may aid people in informing the appropriate relatives about genetic risk.

When a test result is negative, the posttest session may be briefer. It is important, however, to discuss genetic, medical, and psychological implications of a negative result in a family with a known pathogenic variant. For example, it is essential that the person understand that the general population risks for relevant cancer types still apply; additionally, the person’s individual risk of cancer may still be influenced by other risk factors and family history from the other side of the person's family. Furthermore, people may feel distress even when a test is negative. This outcome has been documented in the context of BRCA1/BRCA2 pathogenic variant testing [20] and may also be anticipated in other cancer susceptibility testing. Posttest results discussion of such distress may lead to referral for additional counseling in some cases.

Many individuals benefit from follow-up counseling and consultation with medical specialists after disclosure of genetic test results. This provides an opportunity for further discussion of feelings about their risk statuses, options for risk management (including screening and detection procedures), and implications of the test results for other family members. For example, a standard-of-care randomized controlled trial of 100 female BRCA1/BRCA2 carriers found positive psychological outcomes and improved sleep quality in those who participated in the 12-week Inquiry-Based Stress Reduction (IBSR) intervention. In this study, outcomes were measured 24 to 26 weeks after the IBSR intervention.[21]

### References

Baker DL, Schuette JL, Uhlmann WR, eds.: A Guide to Genetic Counseling. Wiley-Liss, 1998.
Hirschhorn K, Fleisher LD, Godmilow L, et al.: Duty to re-contact. Genet Med 1 (4): 171-2, 1999 May-Jun.11258354
Offit K, Thom P: Ethicolegal aspects of cancer genetics. Cancer Treat Res 155: 1-14, 2010.20517685
Lipkus IM: Numeric, verbal, and visual formats of conveying health risks: suggested best practices and future recommendations. Med Decis Making 27 (5): 696-713, 2007 Sep-Oct.17873259
Ancker JS, Senathirajah Y, Kukafka R, et al.: Design features of graphs in health risk communication: a systematic review. J Am Med Inform Assoc 13 (6): 608-18, 2006 Nov-Dec.16929039
Schapira MM, Nattinger AB, McHorney CA: Frequency or probability? A qualitative study of risk communication formats used in health care. Med Decis Making 21 (6): 459-67, 2001 Nov-Dec.11760103
Ghosh K, Crawford BJ, Pruthi S, et al.: Frequency format diagram and probability chart for breast cancer risk communication: a prospective, randomized trial. BMC Womens Health 8: 18, 2008.18937844
Green MJ, Peterson SK, Baker MW, et al.: Effect of a computer-based decision aid on knowledge, perceptions, and intentions about genetic testing for breast cancer susceptibility: a randomized controlled trial. JAMA 292 (4): 442-52, 2004.15280342
Fransen M, Meertens R, Schrander-Stumpel C: Communication and risk presentation in genetic counseling. Development of a checklist. Patient Educ Couns 61 (1): 126-33, 2006.16406473
Wang C, Gonzalez R, Milliron KJ, et al.: Genetic counseling for BRCA1/2: a randomized controlled trial of two strategies to facilitate the education and counseling process. Am J Med Genet A 134 (1): 66-73, 2005.15690408
Lobb EA, Butow PN, Moore A, et al.: Development of a communication aid to facilitate risk communication in consultations with unaffected women from high risk breast cancer families: a pilot study. J Genet Couns 15 (5): 393-405, 2006.16967332
Mackay J, Schulz P, Rubinelli S, et al.: Online patient education and risk assessment: project OPERA from Cancerbackup. Putting inherited breast cancer risk information into context using argumentation theory. Patient Educ Couns 67 (3): 261-6, 2007.17590305
Green MJ, Peterson SK, Baker MW, et al.: Use of an educational computer program before genetic counseling for breast cancer susceptibility: effects on duration and content of counseling sessions. Genet Med 7 (4): 221-9, 2005.15834239
Coelho JJ, Arnold A, Nayler J, et al.: An assessment of the efficacy of cancer genetic counselling using real-time videoconferencing technology (telemedicine) compared to face-to-face consultations. Eur J Cancer 41 (15): 2257-61, 2005.16176873
Lea DH, Johnson JL, Ellingwood S, et al.: Telegenetics in Maine: Successful clinical and educational service delivery model developed from a 3-year pilot project. Genet Med 7 (1): 21-7, 2005.15654224
Voorwinden JS, Jaspers JP, ter Beest JG, et al.: The introduction of a choice to learn pre-symptomatic DNA test results for BRCA or Lynch syndrome either face-to-face or by letter. Clin Genet 81 (5): 421-9, 2012.22091929
Hall MJ, Manne SL, Winkel G, et al.: Effects of a decision support intervention on decisional conflict associated with microsatellite instability testing. Cancer Epidemiol Biomarkers Prev 20 (2): 249-54, 2011.21212064
Zilliacus EM, Meiser B, Lobb EA, et al.: Are videoconferenced consultations as effective as face-to-face consultations for hereditary breast and ovarian cancer genetic counseling? Genet Med 13 (11): 933-41, 2011.21799430
Forrest LE, Burke J, Bacic S, et al.: Increased genetic counseling support improves communication of genetic information in families. Genet Med 10 (3): 167-72, 2008.18344705
Hamann HA, Smith TW, Smith KR, et al.: Interpersonal responses among sibling dyads tested for BRCA1/BRCA2 gene mutations. Health Psychol 27 (1): 100-9, 2008.18230020
Landau C, Novak AM, Ganz AB, et al.: Effect of Inquiry-Based Stress Reduction on Well-being and Views on Risk-Reducing Surgery Among Women With BRCA Variants in Israel: A Randomized Clinical Trial. JAMA Netw Open 4 (12): e2139670, 2021.34962562

## Cancer Genetics Service Delivery

### Modalities of Genetic Counseling

Cancer risk assessment counseling is a multistep process that traditionally included an in-person pretest and posttest counseling session. In an effort to overcome access barriers, other modalities have been implemented, including group sessions, telephone counseling, and online genetic counseling using remote videoconferencing, which is often referred to as telegenetics.[1-10] Of these other modalities, only telephone counseling has been examined for noninferiority against in-person genetic counseling in a randomized controlled trial.[11-14]

#### Telephone genetic counseling

A systematic review identified 13 published studies that used a randomized controlled trial design to compare pretest and posttest outcomes for in-person genetic counseling with telephone counseling. Knowledge and psychosocial outcomes (e.g., distress) were found to be noninferior, equivalent, or not statistically significant between telephone counseling and in-person counseling. Two studies demonstrated lower testing intention or uptake among participants who received telephone counseling. The majority of studies also found no difference in satisfaction; however, two studies demonstrated higher satisfaction among individuals who received telephone compared with those who received in-person genetic counseling.[14] A subsequent study examined several dimensions of patient perceptions of genetic counseling among participants of a randomized trial of telephone versus in-person genetic counseling.[15] In the 2-week period after their pretest genetic counseling appointment, participants who had telephone-based counseling were more likely to rate it as convenient; however, they also reported lower levels of support and emotional recognition by the counselor. There were no differences in overall satisfaction. Exploratory analysis demonstrated that racial and ethnic minority participants reported lower perceptions of counselor support with in-person counseling when compared with telephone counseling. The opposite was observed for non-Hispanic White participants. Additional studies are needed to confirm these findings given the small sample size. (The studies were conducted prior to the adoption of multigene panel testing.)

Another group reported results of a study in which all participants (N = 1,178) received in-person pretest counseling at one of five participating sites. Those participants willing to be randomized had their results disclosed by telephone (n = 401) or in person (n = 418). Notably, 30% of participants in this study had multigene panel testing. In this trial, telephone disclosure was noninferior to in-person results disclosure when comparing primary psychosocial outcomes (e.g., general and state anxiety). In primary analysis, knowledge did not meet the threshold of noninferiority without imputing missing data. Secondary outcomes related to cancer distress, depression, uncertainty, satisfaction with genetic testing, and behavioral intentions for risk management strategies were not statistically significant between groups.[16]

#### Video-assisted genetic counseling

Studies have also examined the use of online genetic counseling using remote videoconferencing (telegenetics) as an alternative to in-person genetic counseling and demonstrated increases in patient knowledge, high levels of satisfaction, and minimal negative psychosocial outcomes.[17-20]

### Genetic Service Delivery Models

Emerging approaches to delivering clinical genetic services have been examined to facilitate greater access to genetic counseling and testing. These approaches have been utilized to streamline the process by which high-risk or affected individuals are identified and referred to genetic services. These service delivery models vary in the processes by which patients receive genetic education, counseling, and testing, with genetic counseling increasingly taking place only after genetic testing has already occurred.

Several factors have contributed to the provision of genetic testing without pretest genetic counseling. These factors include: (1) expansion of genetic testing criteria, resulting in increased demand for genetic testing; (2) more indications for testing at the time of cancer diagnosis, given that the identification of a pathogenic variant may affect treatment options (e.g., poly [ADP-ribose] polymerase [PARP] inhibitors in BRCA1/BRCA2 positive patients with metastatic human epidermal growth factor receptor 2–negative breast cancer, ovarian cancer, or pancreatic cancer); (3) increasing numbers of patients who undergo tumor genomic testing to guide treatment, which may be followed by confirmatory germline testing; (4) increasing availability of universal testing (e.g., for ovarian, pancreatic, and prostate cancer patients) and consumer-directed genetic testing. Some indications have resulted in patients being offered genetic testing by their health care providers in a nongenetics environment (e.g., by primary care providers [PCP], surgeons, or oncologists), which may then be followed by posttest result interpretation and counseling by the provider or via a genetics specialist.

#### Targeted outreach and testing of high-risk populations

High-risk populations, such as those of Ashkenazi Jewish descent, may be offered genetic testing through targeted outreach and population screening programs without pretest counseling or a streamlined education process that provides written or other materials.[21-25] In an Israeli study that offered population screening via proactive outreach and self-referral, BRCA1/BRCA2 testing uptake was 67%, and satisfaction with the population screening approach was greater than 90% at both 1 week and 6 months posttesting.[21] Posttest genetic counseling was offered in person to BRCA1/BRCA2 carriers with significant family histories of cancer. Letters detailing test results and general screening recommendations were sent to noncarriers with limited family histories. Posttest counseling compliance was 100% for carriers and 87% for noncarriers with suggestive family histories. Notably, gender differences in compliance were found among noncarriers (89% for women vs. 78% for men; P = .01).[21]

A U.S. study deployed community outreach and online interactive pretest education (via a chatbot and video education) for individuals with Ashkenazi Jewish ancestry (i.e., had at least one grandparent who was Ashkenazi Jewish). Participants were then offered genetic testing for the three Ashkenazi Jewish founder pathogenic variants in BRCA1/BRCA2. The study reported a genetic testing uptake rate of 79% among participants.[25] However, only 8% of those who visited the study website enrolled. This suggests that those who enrolled after pretest education were motivated and likely to proceed with genetic testing. Like in the Israeli study, genetic test results were delivered to participants by a clinician (cancer specialist or the participant's PCP) when results were positive or negative and when the participants had an increased risk of carrying a BRCA1/BRCA2 pathogenic variant (based on a familial BRCA1/BRCA2 pathogenic variant or significant family histories of cancer). Negative test results were mailed to all other participants. Of note, participants who tested negative and had significant family histories displayed low adherence to study recommendations for additional genetic testing.

#### Universal germline genetic testing approaches in oncology

Universal germline genetic testing is now standard practice for patients with certain cancers, such as epithelial ovarian, exocrine pancreatic, and metastatic prostate cancers.[26] For more information on hereditary prostate cancer genetic testing, see the Indications for Prostate Cancer Germline Genetic Testing section in Genetics of Prostate Cancer. For more information on hereditary ovarian cancer genetic testing, see the Indications for hereditary breast and gynecologic cancers genetic testing section in Genetics of Breast and Gynecologic Cancers.

Long-standing guidelines for universal germline genetic testing exist for patients with ovarian cancer. National guidelines in the United States [26,27] and international guidelines [28,29] recommend offering genetic testing to all women with ovarian cancer. There are two primary reasons for the endorsement of universal testing in this patient population, given that up to 15% of ovarian cancer patients harbor a pathogenic variant in BRCA1 or BRCA2: (1) to identify patients who may benefit from targeted therapy with a PARP inhibitor, such as olaparib; and (2) to facilitate the identification of at-risk relatives through the process of cascade testing.[26,27,30-32]

In response, various efforts have been made to implement universal germline testing for cancer patients, including embedding genetic services into patients' oncology and oncology-mediated care.[33,34]

##### Embedded genetic services

Studies have examined the impact of embedding a cancer genetic counselor on site at gynecologic oncology clinics to increase referral to genetics and increase the use of genetic counseling among affected women.[33,35-38] Referral rates and genetic counseling uptake improved (up to 85%) following the incorporation of an on-site genetic counselor. Studies reported that patients had shorter appointment visit lengths with the genetic counselor.[35] Patients also had shorter intervals between being referred to the clinic and completing their genetic consultations.[36-38]

##### Oncology-mediated or mainstreamed models of care

Other universal testing efforts have focused on oncology-mediated or mainstreamed models of care wherein oncology physicians provide pretest education and counseling, obtain informed consent, conduct genetic testing, and return negative genetic test results, with possible triaging the return of positive or variants of unknown significance results to genetic counselors.[37,39] One study reported that patients were highly satisfied (>99%) with oncologist-led genetic counseling and testing.[34,39-41]

A systematic review described the results from 11 studies of oncology provider–led germline cancer genetic testing.[34] Most studies (10/11) involved BRCA1/BRCA2 testing in the context of breast or ovarian cancer. Overall, oncologist-led genetic testing resulted in a shorter turnaround time for test results, a higher genetic testing uptake, and similar psychological outcomes when compared with genetic testing conducted via genetic counseling referral. Patients also reported valuing the convenience and continuity of care with a familiar, trusted provider. Patient satisfaction with oncologist-led counseling and testing was high. Oncologists have also reported favorable experiences regarding this counseling approach and find it acceptable.[34,41] However, some studies reported that patients who received pretest genetic counseling by a nongenetics provider were likely to remember fewer elements that were discussed during the informed consent process. Furthermore, some patients did not recall having a pretest informed consent discussion.[34] Other studies have similarly reported that patients learned less and gave less favorable evaluations regarding the helpfulness of the information that they received from oncology-mediated care.[40]

#### Mainstreamed models in primary care

Mainstreaming approaches are also being deployed in non-oncology practices. For example, in a study of five community obstetrics and gynecologic practices, clinicians were trained in hereditary cancer risk assessment. Clinics also modified patient screening practices and workflows. After 8 weeks of deploying the modified workflow, 92.8% (3,811/4,107) of patients were assessed for hereditary cancer risk, and 23.8% (906/3,811) of those assessed met National Comprehensive Cancer Network (NCCN) guidelines for genetic testing. Among those who met NCCN guidelines, 89.7% (813/906) were offered genetic testing by their clinicians. Overall, 26.7% (219/813) of the women provided samples for testing and 20% (165/813) received their results. Satisfaction with the process was high (~97%).[42] Notably, patients who were offered genetic testing during their clinic visits (i.e., point-of-care testing) were more likely to submit a sample (98.1%) than those who were referred to a nurse practitioner to have genetic testing within 2 weeks (40.7%). Results in this study were delivered by the treating clinician.[42]

#### Triaged services using nongenetics providers

Nongenetics providers who receive training in cancer genetics are increasingly using triaged models to increase access to cancer genetics services. These providers may be engaged at different points along the risk assessment, counseling, and testing time line.[43-45] In one example, nurses were trained to provide basic risk assessment and offer BRCA testing to patients in an effort to increase access to genetic service providers in rural settings.[44] Family histories collected via a paper screener administered in mammography or oncology sites were reviewed and triaged by the genetic counselor based on risk status, and subsequent counseling (regarding risk) was provided by either the nurse or the genetic counselor. A fourfold increase in the number of patients seen at the site was observed over a 2-year period. In another study, patient intake workflow was modified to include genetic counseling assistants. In this study, genetic counseling assistants provided pretest education, performed informed consent for testing, and ordered genetic testing for new patients with pancreatic cancer, whereas genetic counselors only reviewed and returned test results.[45] The genetic testing rate increased from 19% to 71% after the clinic began using genetic counseling assistants in their workflow.

### References

Ormond K: Recommendations for telephone counseling. J Genet Couns 9 (1): 63-71, 2000.
Sangha K: Assessment of the effectiveness of genetic counseling by telephone compared to a clinic visit. J Genet Couns 12 (2): 171-84, 2003.
Calzone KA, Prindiville SA, Jourkiv O, et al.: Randomized comparison of group versus individual genetic education and counseling for familial breast and/or ovarian cancer. J Clin Oncol 23 (15): 3455-64, 2005.15908654
Jenkins J, Calzone KA, Dimond E, et al.: Randomized comparison of phone versus in-person BRCA1/2 predisposition genetic test result disclosure counseling. Genet Med 9 (8): 487-95, 2007.17700386
Peshkin BN, Demarco TA, Graves KD, et al.: Telephone genetic counseling for high-risk women undergoing BRCA1 and BRCA2 testing: rationale and development of a randomized controlled trial. Genet Test 12 (1): 37-52, 2008.18373403
Zilliacus EM, Meiser B, Lobb EA, et al.: Women's experience of telehealth cancer genetic counseling. J Genet Couns 19 (5): 463-72, 2010.20411313
Rothwell E, Kohlmann W, Jasperson K, et al.: Patient outcomes associated with group and individual genetic counseling formats. Fam Cancer 11 (1): 97-106, 2012.22057473
Platten U, Rantala J, Lindblom A, et al.: The use of telephone in genetic counseling versus in-person counseling: a randomized study on counselees' outcome. Fam Cancer 11 (3): 371-9, 2012.22399327
Benusiglio PR, Di Maria M, Dorling L, et al.: Hereditary breast and ovarian cancer: successful systematic implementation of a group approach to genetic counselling. Fam Cancer 16 (1): 51-56, 2017.27624814
Fournier DM, Bazzell AF, Dains JE: Comparing Outcomes of Genetic Counseling Options in Breast and Ovarian Cancer: An Integrative Review . Oncol Nurs Forum 45 (1): 96-105, 2018.29251290
Schwartz MD, Valdimarsdottir HB, Peshkin BN, et al.: Randomized noninferiority trial of telephone versus in-person genetic counseling for hereditary breast and ovarian cancer. J Clin Oncol 32 (7): 618-26, 2014.24449235
Kinney AY, Steffen LE, Brumbach BH, et al.: Randomized Noninferiority Trial of Telephone Delivery of BRCA1/2 Genetic Counseling Compared With In-Person Counseling: 1-Year Follow-Up. J Clin Oncol 34 (24): 2914-24, 2016.27325848
Kinney AY, Butler KM, Schwartz MD, et al.: Expanding access to BRCA1/2 genetic counseling with telephone delivery: a cluster randomized trial. J Natl Cancer Inst 106 (12): , 2014.25376862
Athens BA, Caldwell SL, Umstead KL, et al.: A Systematic Review of Randomized Controlled Trials to Assess Outcomes of Genetic Counseling. J Genet Couns 26 (5): 902-933, 2017.28255928
Peshkin BN, Kelly S, Nusbaum RH, et al.: Patient Perceptions of Telephone vs. In-Person BRCA1/BRCA2 Genetic Counseling. J Genet Couns 25 (3): 472-82, 2016.26455498
Bradbury AR, Patrick-Miller LJ, Egleston BL, et al.: Randomized Noninferiority Trial of Telephone vs In-Person Disclosure of Germline Cancer Genetic Test Results. J Natl Cancer Inst 110 (9): 985-993, 2018.29490071
Otten E, Birnie E, Ranchor AV, et al.: Telegenetics use in presymptomatic genetic counselling: patient evaluations on satisfaction and quality of care. Eur J Hum Genet 24 (4): 513-20, 2016.26173963
Buchanan AH, Datta SK, Skinner CS, et al.: Randomized Trial of Telegenetics vs. In-Person Cancer Genetic Counseling: Cost, Patient Satisfaction and Attendance. J Genet Couns 24 (6): 961-70, 2015.25833335
Bradbury A, Patrick-Miller L, Harris D, et al.: Utilizing Remote Real-Time Videoconferencing to Expand Access to Cancer Genetic Services in Community Practices: A Multicenter Feasibility Study. J Med Internet Res 18 (2): e23, 2016.26831751
Solomons NM, Lamb AE, Lucas FL, et al.: Examination of the Patient-Focused Impact of Cancer Telegenetics Among a Rural Population: Comparison with Traditional In-Person Services. Telemed J E Health 24 (2): 130-138, 2018.28737998
Lieberman S, Tomer A, Ben-Chetrit A, et al.: Population screening for BRCA1/BRCA2 founder mutations in Ashkenazi Jews: proactive recruitment compared with self-referral. Genet Med 19 (7): 754-762, 2017.27929526
Metcalfe KA, Poll A, Royer R, et al.: Screening for founder mutations in BRCA1 and BRCA2 in unselected Jewish women. J Clin Oncol 28 (3): 387-91, 2010.20008623
Metcalfe KA, Mian N, Enmore M, et al.: Long-term follow-up of Jewish women with a BRCA1 and BRCA2 mutation who underwent population genetic screening. Breast Cancer Res Treat 133 (2): 735-40, 2012.22240989
Gronwald J, Huzarski T, Byrski T, et al.: Direct-to-patient BRCA1 testing: the Twoj Styl experience. Breast Cancer Res Treat 100 (3): 239-45, 2006.16807675
Morgan KM, Hamilton JG, Symecko H, et al.: Targeted BRCA1/2 population screening among Ashkenazi Jewish individuals using a web-enabled medical model: An observational cohort study. Genet Med 24 (3): 564-575, 2022.34906490
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 2.2024. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed September 18, 2024.
Society of Gynecologic Oncology: SGO Clinical Practice Statement: Genetic Testing for Ovarian Cancer. 2014. Available online (https://www.sgo.org/clinical-practice/guidelines/genetic-testing-for-ovarian-cancer/). Last accessed December 9, 2024.
Marth C, Hubalek M, Petru E, et al.: AGO Austria recommendations for genetic testing of patients with ovarian cancer. Wien Klin Wochenschr 127 (15-16): 652-4, 2015.26109557
Vergote I, Banerjee S, Gerdes AM, et al.: Current perspectives on recommendations for BRCA genetic testing in ovarian cancer patients. Eur J Cancer 69: 127-134, 2016.27821315
McCuaig JM, Stockley TL, Shaw P, et al.: Evolution of genetic assessment for BRCA-associated gynaecologic malignancies: a Canadian multisociety roadmap. J Med Genet 55 (9): 571-577, 2018.30042185
Zhang S, Royer R, Li S, et al.: Frequencies of BRCA1 and BRCA2 mutations among 1,342 unselected patients with invasive ovarian cancer. Gynecol Oncol 121 (2): 353-7, 2011.21324516
Kurian AW, Ward KC, Howlader N, et al.: Genetic Testing and Results in a Population-Based Cohort of Breast Cancer Patients and Ovarian Cancer Patients. J Clin Oncol 37 (15): 1305-1315, 2019.30964716
Lin J, Sharaf RN, Saganty R, et al.: Achieving universal genetic assessment for women with ovarian cancer: Are we there yet? A systematic review and meta-analysis. Gynecol Oncol 162 (2): 506-516, 2021.34023131
Scheinberg T, Young A, Woo H, et al.: Mainstream consent programs for genetic counseling in cancer patients: A systematic review. Asia Pac J Clin Oncol 17 (3): 163-177, 2021.32309911
Kentwell M, Dow E, Antill Y, et al.: Mainstreaming cancer genetics: A model integrating germline BRCA testing into routine ovarian cancer clinics. Gynecol Oncol 145 (1): 130-136, 2017.28162234
Senter L, O'Malley DM, Backes FJ, et al.: Genetic consultation embedded in a gynecologic oncology clinic improves compliance with guideline-based care. Gynecol Oncol 147 (1): 110-114, 2017.28800943
Bednar EM, Oakley HD, Sun CC, et al.: A universal genetic testing initiative for patients with high-grade, non-mucinous epithelial ovarian cancer and the implications for cancer treatment. Gynecol Oncol 146 (2): 399-404, 2017.28610746
Rana HQ, Kipnis L, Hehir K, et al.: Embedding a genetic counselor into oncology clinics improves testing rates and timeliness for women with ovarian cancer. Gynecol Oncol 160 (2): 457-463, 2021.33229043
Colombo N, Huang G, Scambia G, et al.: Evaluation of a Streamlined Oncologist-Led BRCA Mutation Testing and Counseling Model for Patients With Ovarian Cancer. J Clin Oncol 36 (13): 1300-1307, 2018.29558274
McCuaig JM, Thain E, Malcolmson J, et al.: A Comparison of Patient-Reported Outcomes Following Consent for Genetic Testing Using an Oncologist- or Genetic Counselor-Mediated Model of Care. Curr Oncol 28 (2): 1459-1471, 2021.33917963
Richardson M, Min HJ, Hong Q, et al.: Oncology Clinic-Based Hereditary Cancer Genetic Testing in a Population-Based Health Care System. Cancers (Basel) 12 (2): , 2020.32028617
DeFrancesco MS, Waldman RN, Pearlstone MM, et al.: Hereditary Cancer Risk Assessment and Genetic Testing in the Community-Practice Setting. Obstet Gynecol 132 (5): 1121-1129, 2018.30303907
DeTroye A, Gabbett K, Yi C, et al.: Genetic testing for patients at risk of hereditary breast and ovarian cancer. JAAPA 35 (10): 48-52, 2022.36165549
Cohen SA, Nixon DM: A collaborative approach to cancer risk assessment services using genetic counselor extenders in a multi-system community hospital. Breast Cancer Res Treat 159 (3): 527-34, 2016.27581128
Walker EJ, Goldberg D, Gordon KM, et al.: Implementation of an Embedded In-Clinic Genetic Testing Station to Optimize Germline Testing for Patients with Pancreatic Adenocarcinoma. Oncologist 26 (11): e1982-e1991, 2021.34506673

## Ethical, Legal, and Social Implications

### Duty to Warn: Considerations About Providers’ Disclosure of Patient’s Genetic Information to At-Risk Relatives

The identification of hereditary cancer risks in patients, through a pedigree-based approach, clinical diagnosis, and/or the results of genetic testing, has implications for both patients and their biological family members. One of the major components of genetic counseling, as recommended by many professional medical societies, is to inform patients about familial risk and to encourage discussion with relatives.[1-6] For more information about disclosing genetic test results to relatives, see the Strategies to facilitate cascade genetic testing section or the Family communication about genetic testing and hereditary risk section in Genetics of Breast and Gynecologic Cancers.

When patients do not inform their at-risk relatives about potentially actionable genetic risks (e.g., pathogenic variants in high-risk genes such as BRCA1 or BRCA2) or do not give their providers permission to share these results, providers may face a dilemma about their duty to warn the relatives. There are several ethical and legal considerations that factor into decisions about what responsibility, if any, providers have to directly inform at-risk relatives about hereditary cancer risks.

If a provider is considering overriding patient confidentiality or consent to directly notify relatives about genetic information, it is important to consider a consultation with one or more of the following: ethicist, ethics committee, legal counsel, privacy officer, and, if applicable, institutional review board to assure adherence to local ethical standards and legal, regulatory, and privacy requirements.

#### Duty to warn considerations

Patients are encouraged to provide at-risk relatives with genetic testing results that reveal pathogenic or likely pathogenic variants. This is especially encouraged when patients have moderate-to-high risk variants that are associated with increased cancer risk and may guide decisions about cancer screening and risk reduction behaviors.

If a patient with a pathogenic variant declines to notify at-risk relatives, there is debate about whether his/her health care provider has a duty to warn these family members.[7] The concept of duty to warn has sparked much discussion in the medical community. This issue has been examined from legal and ethical perspectives. Medical organizations have also published expert opinions on a provider's duty to warn at-risk relatives. For example, the American Society of Human Genetics (ASHG) outlined circumstances in which it could be permissible for a health care provider to consider directly contacting and notifying at-risk relatives.[5] (The ASHG statement mentioned above was published in 1998, prior to the publication of HIPAA's Privacy Rule. This ASHG statement has not been updated since.) Such circumstances may include the following:[5]

1. There is a high likelihood of harm if relatives are not warned.
2. The threat of disease risk is foreseeable and imminent.
3. The disease or condition is preventable or treatable.
4. The patient, despite encouragement, refuses to inform family members.
5. The harm of nondisclosure is greater than the harm of disclosure.
6. The at-risk relative(s) are identifiable and may include first-, second-, and third-degree relatives.

It is uncommon for providers to breach a patient's confidentiality by informing at-risk relatives about a genetic test result.

It is possible that the patient refuses to inform family members but gives permission for their provider to directly contact their at-risk relatives. In such instances, it is important to document the patient’s consent and consider the optimum methods for communicating with relatives, as well as the provider’s resources to follow-up with such requests.[8] In addition, even when the patient consents to the provider contacting relatives directly, it is important to consider a consultation with one or more of the following: ethicist, ethics committee, legal counsel, privacy officer, and, if applicable, institutional review board to assure adherence to local ethical standards and legal, regulatory, and privacy requirements.

Many providers may not know the identity of at-risk relatives. Providers also may not be able to obtain or confirm a relative's contact information if it was obtained from publicly available resources. Thus, duty to warn dilemmas arise most frequently when a provider or a provider's medical system treats more than one individual from the same family or when a provider has already had contact with a patient's family members.

For more information about informing at-risk relatives, see the Strategies to facilitate cascade genetic testing section or the Family communication about genetic testing and hereditary risk section in Genetics of Breast and Gynecologic Cancers.

#### Court holdings regarding duty to warn

There are very few legal precedents that guide whether the duty to directly warn family members is the responsibility of the patient or the provider. The two most prominent cases related to hereditary cancer risk, Pate v Threlkel (regarding medullary thyroid cancer) and Safer v Pack (regarding familial adenomatous polyposis), are also dated (1995 and 1996, respectively) and may have the most relevance only in the states in which the cases were adjudicated (Florida and New Jersey, respectively).[9,10] These cases and the potential implications of their holdings are discussed elsewhere.[11-15]

#### Guidelines and legal/legislative frameworks regarding duty to warn

In deciding whether there may be a duty to warn at-risk relatives about hereditary risk, it is important to balance the bioethical constructs of beneficence and nonmaleficence (providing benefit and avoiding harm, respectively) and autonomy with other factors such as professional societies’ recommendations, state and federal legislation, and court holdings from various states. The definition of genetic information (related to hereditary risk) may vary depending on the legal case and the language used in state and federal legislation, although it generally encompasses genetic testing, as well as family history information. The information below pertains to guidance in the United States, as there is variability in international perspectives and policies.[16-19]

##### Professional society guidelines regarding duty to warn

Many professional medical societies and government agencies have published their positions and recommendations on communication between a health care provider and a patient's relatives in regard to disclosure of genetic risk. Several organizations such as the American Medical Association (https://www.ama-assn.org), American Society of Clinical Oncology (https://www.asco.org/), National Society of Genetic Counselors (https://www.nsgc.org/), and the International Society of Nurses in Genetics (https://www.isong.org/) recommend that patients who undergo genetic testing disclose the information directly to their at-risk relatives and do not recommend provider notification of relatives without consent. However, the American Society of Human Genetics, which encourages individuals to notify their relatives directly, also provides an explication for criteria where it may be ethically permissible for providers to directly notify at-risk relatives.[5]

#### Federal and state laws regarding duty to warn

At the federal level, strict nondisclosure policies govern private health information.[7,11] The Health Insurance Portability and Accountability Act (HIPAA) applies to protected health information in living and deceased individuals.[20] Specifically, the Standards for Privacy of Individually Identifiable Health Information (Privacy Rule, in effect since 2003), states that it is permissible to disclose health information without consent when the public interest is at risk;[21,22] therefore, under certain conditions, exceptions to the nondisclosure policy include the following:

1. There is serious or imminent threat to the health or safety of a person or the public.
2. The threat constitutes an imminent, serious threat to an identifiable third party.
3. The physician has the capacity to avert significant harm.

In addition, HIPAA contains a minimum necessary standard, which means that entities that are subject to such regulations can only request and receive information relevant to a specific purpose.[7,23] The type and extent of genetic information that can be released to relatives depends on several factors. These factors include why the genetic data were obtained (i.e., for research purposes or for public health purposes) and if the genetic data have the potential to support medical decision making for cancer treatment.[7,23] For example, in some instances it may be permissible for the physician of a genetically tested patient to share results with a relative’s physician if they are relevant to the relative's management recommendations.[23] The interpretation of this standard relates to disclosure to another provider, not the at-risk relatives directly.

At the state level, there is significant variability in statutes as they relate to genetic privacy and when, how, by, and to whom genetic information can be released.[7] The National Human Genome Research Institute at the National Institutes of Health maintains the Genome Statute and Legislative Database (https://www.genome.gov/about-genomics/policy-issues/Genome-Statute-Legislation-Database), which is updated regularly.

If there is a question about whether it is appropriate to breach patient confidentiality to warn relatives, it is important to review these regulations, as well as federal and case law with an ethicist, ethics committee, legal counsel, and/or privacy officer to ensure adherence to local ethical standards and legal, regulatory, and privacy requirements.

#### Duty to warn considerations in deceased individuals

The section above primarily addresses the duty to warn relatives when a living patient is unwilling to do so. However, concerns also exist about disclosure of genetic testing results from deceased individuals. This concern has arisen in research contexts related to targeted research findings (i.e., findings directly related to the study at hand) or secondary findings, in biobanks, and in clinical contexts.[24-27] Pragmatic tools for returning research results are available elsewhere.[28]

In clinical practice, the duty to warn about genetic testing results in a deceased individual has arisen after such testing is performed as part of an autopsy (e.g., revealing an inherited cause for sudden cardiac death).[29,30] However, in the clinical oncology setting, the question about providers disclosing a decedent’s test result to at-risk relatives may occur in several contexts. Examples include the following:

1. When cancer patients die before germline genetic testing results became available or before results were disclosed to them, and the result is positive for a pathogenic or likely pathogenic variant in a high-risk gene such as TP53, BRCA1, BRCA2, or those associated with Lynch syndrome.
2. When a variant of uncertain significance is upgraded to a likely or known pathogenic variant, and the patient was not alive to receive the updated information.
3. When at-risk relatives request the decedent’s testing result to make more informed testing decisions for themselves.

In anticipation of these possible scenarios, some genetics providers may ask patients to sign a form designating which individuals can access their genetic testing results.[28,31] This form can specify whether this disclosure can occur after death, regardless of whether the patient had received the results. The form contains the relatives’ full names, relationships to the patient, postal addresses, and if possible, mobile phone numbers and email addresses. NCCN recommends discussing the release of genetic test results to relatives during pretest counseling in the event that the patient dies or becomes incapacitated.[32]

HIPAA is a federal law that applies to protected health information in living and deceased individuals.[20] Unless the deceased individual had expressly stated that genetic testing results should not be shared, under HIPAA, after all relevant points of the law have been considered, it may be possible that this information could be shared with relatives.[20,33]

It is important to contact a privacy officer or a legal counsel before disclosing a deceased individual's test results to relatives. Privacy officers can determine if documentation is required (e.g., demonstrating who the personal representative is/was for the decedent), if specific regulations apply, and if the deceased individual provided permission to release and/or share genetic test results. In addition, an ethicist, an ethics committee, and, if applicable, an institutional review board may be consulted to ensure adherence to local ethical standards and legal, regulatory, and privacy requirements.

#### Duty to warn versus duty to rescue

Traditionally, duty to warn refers to a provider's potential responsibility to notify a patient’s at-risk biological relatives, such as children and siblings, about a serious hereditary risk. However, more recently, questions have arisen about the duty to warn or duty to rescue the person being tested on the basis of the identification of secondary genomic findings, or genomic testing results that are potentially actionable but were not sought out as part of the indication for testing.[34]

For example, the American College of Medical Genetics and Genomics (ACMG) recommends that pathogenic variants in 73 genes (https://www.ncbi.nlm.nih.gov/clinvar/docs/acmg/), including 28 genes associated with 16 cancer/neoplastic syndromes should be reported any time an adult or child undergoes clinical genomic sequencing, regardless of the indication.[35-38] In 2019, the ACMG clarified its position, noting that the list of secondary findings genes was not intended or validated for use in population screening.[39] However, ACMG's working groups are exploring which genetic variants are the most important to disclose to asymptomatic individuals.[35]

The ACMG also recommends that individuals undergo an informed consent process which allows them to opt out of receiving secondary findings.[40,41] Of note, various clinical programs, research programs, and laboratories have devised their own list of genes in which identified pathogenic variants could be released as secondary findings (for more information, see [42] [eMERGE] and [43] [MyCode/Geisinger]). In many cases, these gene lists are much broader than the one recommended by ACMG. ACMG's secondary findings list does not include several high-to-moderate cancer risk genes for which screening and risk-reduction measures may be recommended.[32,44]

However, for many of the genes on the ACMG list, the ACMG and others acknowledge the potential uncertainty about penetrance and, therefore, recommended medical management for individuals who test positive without relevant personal or (known) family history.[35,39] This consideration may add to the complexity of patient-provider decision making about expanding genetic testing to at-risk relatives.

In light of the complexities associated with possible outcomes of genomic sequencing, approaches to consenting patients about the types of results they would like to receive may include a discussion of the range of potential findings as opposed to a description of the medical implications for pathogenic variants in a host of specific genes.[45,46]

For example, pathogenic variants may be classified as medically actionable, such as those identified in BRCA1/BRCA2 or MSH2. Other variants may be clinically valid but are associated with a range of risk; these variants may have clinical utility limited to specific circumstances, including the following:

- Some genetic variants may be associated with modest increases in cancer risk.
- Pharmacogenomic variants generally do not predict disease risk but have clinical utility for individuals exposed to certain medications.
- Some variants may reveal an individual's carrier status for Mendelian conditions. These results may not be relevant for patients who do not have children or do not plan to have children. However, these results can have reproductive implications for relatives.
- Highly penetrant risk variants may be identified for which few options exist to lessen disease course or risk (e.g., for amyotrophic lateral sclerosis/Lou Gehrig’s disease or early onset Alzheimer disease).[46]

Another consideration is that somatic testing of tumors may reveal pathogenic variants that, if confirmed in the germline, may have implications for both the patient tested (e.g., with respect to systemic treatment of the current cancer and risks for other cancers) and his or her relatives.[47-50] This concern may also arise in the context of immunohistochemistry (IHC) or microsatellite instability (MSI) testing of colorectal cancer or uterine tumors, in which testing may be performed primarily to guide treatment of the patient, but subsequent germline testing may also determine whether the patient is affected with Lynch syndrome.[51,52] Considerations about the implications for relatives and the potential benefits of cascade testing in reducing morbidity and mortality from Lynch syndrome are particularly relevant given that universal testing of colorectal and uterine tumors is increasingly performed at the time of diagnosis, which may include tumor sequencing instead of IHC or MSI screening.[53,54] Thus, tests performed on tumor tissue, particularly when followed by confirmatory germline testing, may raise dual concerns about the duty to rescue (the patient) and a possible duty to warn at-risk relatives. One way to address these concerns is to have patients undergo an informed consent process before any tumor testing to alert them about the importance and implications of germline testing for themselves and their relatives.[55-57] For more information, see the Duty to warn considerations section.

### Employment and Insurance Discrimination

Genetic information obtained from genetic susceptibility tests may have medical, economic, and psychosocial implications for the individual tested and his or her family members. The potential for employment and insurance discrimination is a common concern for individuals considering genetic testing.[58-61] However, there is limited documentation of employment and insurance discrimination on the basis of hereditary cancer genetic testing results. For more information on discrimination associated with hereditary cancer genetic testing, see the Informed Consent section.

#### Legal proceedings, federal/state legislation, and recommendations of professional organizations regarding employment and insurance discrimination

State and federal legislation statutes have been developed to prevent the use of genetic information for employment practices, such as hiring, promotion, and salary decisions; and insurance policies, including life and health coverage, by employers, schools, government agencies, and insurers.[62] According to Executive Order 13145 (https://www.transportation.gov/sites/dot.gov/files/docs/eo13145_0_0.pdf), federal departments and agencies are prohibited from discriminating against employees on the basis of genetic test results or information about a request for genetic testing services.[63] Employers and insurers are prohibited from intentionally lowering policy rates by using practices such as screening for individuals who are at risk of becoming ill or dying because of genetic disease susceptibility, such as cancer.[63] These provisions were extended by the Genetic Information Nondiscrimination Act (GINA) in 2008. For more information, see the GINA section. Federal laws, including GINA, do not cover employer-provided life and disability insurance; however, some states do have legislation addressing the use of genetic information for life and disability policies. Current state statutes and bills may be found through NHGRI's Genome Statute and Legislation Database (https://www.genome.gov/about-genomics/policy-issues/Genome-Statute-Legislation-Database), which is a useful resource for patients to consult before undergoing genetic testing. Examples of relevant legislation regarding genetic information are summarized in Table 2. The information in this table is not comprehensive but provides key points only. See the original sources for more information.

Table 2. Comparison of Federal Legislation Addressing Genetic Coverage, Limitations, and Protections^a^

Law | Coverage Examples | Key Limitations | Protects All Americans?
Civil Rights Act of 1964 (https://www.eeoc.gov/laws/statutes/titlevii.cfm) | Employment only | Does not apply to health insurance | Yes
Civil Rights Act of 1964 (https://www.eeoc.gov/laws/statutes/titlevii.cfm) | Applies in instances of discrimination based on genetic information if associated with race or ethnic groups | Strong association with a racial or ethnic group for hereditary cancers is rare | Yes
Americans with Disabilities Act of 1990 (https://www.eeoc.gov/americans-disabilities-act-1990-original-text) | Disabilities associated with manifesting genetic information | Does not apply to health insurance | Yes
Health Insurance Portability and Accountability Act of 1996 (https://www.hhs.gov/hipaa/index.html) | Group health insurance plans | Does not stop insurers from requiring genetic tests | Yes
Health Insurance Portability and Accountability Act of 1996 (https://www.hhs.gov/hipaa/index.html) | Group health insurance plans | Genetic information is not defined | Yes
Health Insurance Portability and Accountability Act of 1996 (https://www.hhs.gov/hipaa/index.html) | Forbids excluding an individual in a group health plan due to genetic information | Genetic information can be used for plan underwriting | Yes
Health Insurance Portability and Accountability Act of 1996 (https://www.hhs.gov/hipaa/index.html) | Forbids premium increases for different group plan members | Disclosure of genetic information is not restricted | Yes
Health Insurance Portability and Accountability Act of 1996 (https://www.hhs.gov/hipaa/index.html) | Preexisting conditions cannot include predictive genetic information | Does not apply to individual health plans, unless covered by the portability provision | Yes
Executive Order 13145 of 2000 (https://www.eeoc.gov/history/executive-order-13145-prohibit-discrimination-federal-employment-based-genetic-information) | Forbids federal employee workplace genetic discrimination | Does not apply to health insurance | No; excludes members of the United States military and anyone who is NOT a federal employee
Executive Order 13145 of 2000 (https://www.eeoc.gov/history/executive-order-13145-prohibit-discrimination-federal-employment-based-genetic-information) | Forbids federal employee workplace genetic discrimination | Only applies to federal employees | No; excludes members of the United States military and anyone who is NOT a federal employee
Genetic Information Nondiscrimination Act of 2008 (GINA) (Enacted in 2009) (https://www.govinfo.gov/content/pkg/PLAW-110publ233/pdf/PLAW-110publ233.pdf) | Forbids genetic discrimination in the workplace and in health insurance | Civil suit is restricted to only those who have had all administrative remedies exhausted | No; excludes members of the United States military, veterans obtaining health care through the Veteran’s Administration, and the Indian Health Service
Genetic Information Nondiscrimination Act of 2008 (GINA) (Enacted in 2009) (https://www.govinfo.gov/content/pkg/PLAW-110publ233/pdf/PLAW-110publ233.pdf) | Genetic information broadly defined | Civil suit is restricted to only those who have had all administrative remedies exhausted | No; excludes members of the United States military, veterans obtaining health care through the Veteran’s Administration, and the Indian Health Service
Genetic Information Nondiscrimination Act of 2008 (GINA) (Enacted in 2009) (https://www.govinfo.gov/content/pkg/PLAW-110publ233/pdf/PLAW-110publ233.pdf) | Specific to group and individual insurance plans | Civil suit is restricted to only those who have had all administrative remedies exhausted | No; excludes members of the United States military, veterans obtaining health care through the Veteran’s Administration, and the Indian Health Service
Genetic Information Nondiscrimination Act of 2008 (GINA) (Enacted in 2009) (https://www.govinfo.gov/content/pkg/PLAW-110publ233/pdf/PLAW-110publ233.pdf) | Forbids use of genetic information in underwriting | Civil suit is restricted to only those who have had all administrative remedies exhausted | No; excludes members of the United States military, veterans obtaining health care through the Veteran’s Administration, and the Indian Health Service
Genetic Information Nondiscrimination Act of 2008 (GINA) (Enacted in 2009) (https://www.govinfo.gov/content/pkg/PLAW-110publ233/pdf/PLAW-110publ233.pdf) | Forbids requiring genetic testing by employers and insurers | Does not cover life, disability, and long-term care insurance | No; excludes members of the United States military, veterans obtaining health care through the Veteran’s Administration, and the Indian Health Service
Patient Protection and Affordable Care Act (ACA) (Enacted in 2010) (https://www.hhs.gov/healthcare/about-the-aca/index.html) | Group or individual health insurance issuers must provide coverage for all individuals who request it | Health plans can set coverage limits on services that are not considered essential | Yes
Patient Protection and Affordable Care Act (ACA) (Enacted in 2010) (https://www.hhs.gov/healthcare/about-the-aca/index.html) | Eliminates preexisting coverage as a reason to exclude coverage | Screening and preventive medicine coverage have some restrictions | Yes
Patient Protection and Affordable Care Act (ACA) (Enacted in 2010) (https://www.hhs.gov/healthcare/about-the-aca/index.html) | Eliminates annual and lifetime caps on insurance coverage | Genetic counseling and testing coverage does not apply to everyone (e.g., it does not cover men, Lynch syndrome testing, or women who do not meet USPSTF guidelines for BRCA1/BRCA2 testing (https://www.uspreventiveservicestaskforce.org/uspstf/recommendation/brca-related-cancer-risk-assessment-genetic-counseling-and-genetic-testing)) | Yes
Patient Protection and Affordable Care Act (ACA) (Enacted in 2010) (https://www.hhs.gov/healthcare/about-the-aca/index.html) | Caps out-of-pocket costs for health care | | Yes
Patient Protection and Affordable Care Act (ACA) (Enacted in 2010) (https://www.hhs.gov/healthcare/about-the-aca/index.html) | Covers, without a copayment, some cancer screening and preventive services | | Yes
Patient Protection and Affordable Care Act (ACA) (Enacted in 2010) (https://www.hhs.gov/healthcare/about-the-aca/index.html) | Covers genetic counseling and BRCA1/BRCA2 testing for women who meet certain criteria | | Yes

USPSTF = United States Preventive Services Task Force.

^a^Adapted from Leib et al.,[64] NHGRI,[65] and FORCE.[66]

##### Genetic Information Nondiscrimination Act of 2008 (GINA)

This U.S. federal law contains many protections against discrimination based on genetic information.[67-70] Examples of specific provisions are as follows:

- Prohibits access to individuals’ personal genetic information by insurance companies and by employers.
- Prohibits insurance companies from requesting that applicants for group or individual health coverage plans be subjected to genetic testing or screening and prohibits them from discriminating against health plan applicants based on individual genetic information.
- Prohibits employers from using genetic information to refuse employment and prohibits them from collecting employees’ personal genetic information without their explicit consent.
- Prohibits employment agencies from failing or refusing to refer a candidate on the basis of genetic information.[67]
- Prohibits labor organizations from refusing membership on the basis of a member's genetic make-up.[67]
- Does not mandate coverage for medical tests or treatments.[68]
- Does not prohibit medical underwriting based on current health status.[68]
- Does not limit a treating health provider, including those employed by or affiliated with health plans, from requesting or notifying individuals about genetic tests.[69]
- Does not prohibit occupational testing for toxic monitoring programs, employer-sponsored wellness programs, administration of federal and state family and medical leave laws, and certain cases of inadvertent acquisition of genetic information.[70]

GINA amends and/or extends coverage of HIPAA, ADA, and the Employee Retirement Income Security Act by including genetic information under medical privacy and confidentiality legislation, and employment and insurance determinations. Additionally, with the passage of GINA, researchers and clinicians can encourage participation in clinical trials and appropriate genetic testing knowing that there are federal protections against discrimination based on the results of genetic testing. GINA established the minimum protection level that must be met in all states. However, for states with more robust legislation in place, GINA does not weaken existing protections provided by state law.

However, GINA has several limitations, including the following:

1. GINA does not apply to members of the United States military, to veterans obtaining health care through the Veteran’s Administration, or to the Indian Health Service because the laws amended by GINA do not apply to these groups and programs.
2. The legislation does not apply to life insurance, long-term care insurance, or disability insurance. Even though GINA does not provide protection for employer-provided disability and life insurance, some states do encompass these arenas in addition to employment, genetic privacy, health insurance, health insurance enforcement, life, disability, and long-term care. NHGRI's Genome Statute and Legislation Database (https://www.genome.gov/about-genomics/policy-issues/Genome-Statute-Legislation-Database) provides a searchable listing of state statutes and bills related to the following topics: direct-to-consumer genetic testing, employment and insurance nondiscrimination, health insurance coverage, privacy, research, and the use of residual newborn screening specimens.
3. GINA’s employment provisions generally do not apply to employers with fewer than 15 employees.[68]

Under GINA, it is permissible for employers to request employees' genetic information for the purposes of voluntary wellness programs. However, employers cannot encourage employees to provide their genetic information; this means that if an employee chooses to give genetic information to the wellness program, they cannot receive an additional reward for doing so. Conversely, if an employee chooses to withhold genetic information, they cannot be penalized.[65] Regulations regarding workplace wellness programs have been amended by the U.S. Equal Employment Opportunity Commission, and they are in the process of further revision.[71] Thus, before providing genetic information to such wellness programs, patients should be informed about current regulations and provisions for privacy and confidentiality.

##### Exception to protections against employment and insurance discrimination: Military personnel

GINA and other state and federal protections do not extend to genetic testing of active duty military personnel or genetic information obtained from active duty military personnel.[72] In the military, genetic testing provides medical information that is to be used to protect military personnel from potentially harmful duties or exposures that could stimulate or aggravate a health problem. For example, use of certain antimalaria medications in individuals with glucose 6-phosphate dehydrogenase deficiency can result in red blood cell rupture. Therefore, some genetic information may be critical for maintaining the health and safety of military personnel, given the possible stressful occupational environments they may face. In addition, all military personnel provide a DNA sample to be maintained in a repository that can be used for identification purposes.[73]

Results of genetic tests for disease predisposition could influence military eligibility for new enlistments. For current military personnel, genetic test results could influence worldwide eligibility, assignments, and promotions.

Thus, it is important for individuals who are considering enlisting in the military or those who are active duty to determine what specific policies apply to them, and what the implications of genetic testing may be for their current and future military career.[59] In addition, they should be aware of the potential implications of clinical and research genetic testing and possible concerns related to direct-to-consumer genomic testing.[74]

### References

Robson ME, Storm CD, Weitzel J, et al.: American Society of Clinical Oncology policy statement update: genetic and genomic testing for cancer susceptibility. J Clin Oncol 28 (5): 893-901, 2010.20065170
Robson ME, Bradbury AR, Arun B, et al.: American Society of Clinical Oncology Policy Statement Update: Genetic and Genomic Testing for Cancer Susceptibility. J Clin Oncol 33 (31): 3660-7, 2015.26324357
National Society of Genetic Counselors: National Society of Genetic Counselors Code of Ethics. Chicago, Il: National Society of Genetic Counselors, 2006. Also available online (https://www.nsgc.org/Policy-Research-and-Publications/Code-of-Ethics-Conflict-of-Interest). Last accessed December 9, 2024.
International Society of Nurses in Genetics: Brief Statement of Need/Importance: Privacy and Confidentiality of Genetic Information: The Role of the Nurse. Pittsburgh, Pa: International Society of Nurses in Genetics, 2018. Also available online (https://www.isong.org/resources/Documents/ISONG%20Position%20Statement_Privacy%20and%20Confidentiality%20of%20Genetic%20Information%20approved%20May%201%202018.pdf). Last accessed December 9, 2024.
ASHG statement. Professional disclosure of familial genetic information. The American Society of Human Genetics Social Issues Subcommittee on Familial Disclosure. Am J Hum Genet 62 (2): 474-83, 1998.9537923 98196478
Burke W, Press N: Genetics as a tool to improve cancer outcomes: ethics and policy. Nat Rev Cancer 6 (6): 476-82, 2006.16723994
Clayton EW, Evans BJ, Hazel JW, et al.: The law of genetic privacy: applications, implications, and limitations. J Law Biosci 6 (1): 1-36, 2019.31666963
Roberts MC, Dotson WD, DeVore CS, et al.: Delivery Of Cascade Screening For Hereditary Conditions: A Scoping Review Of The Literature. Health Aff (Millwood) 37 (5): 801-808, 2018.29733730
Florida. Supreme Court: Pate v. Threlkel. Wests South Report 661: 278-82, 1995.12041297
New Jersey. Superior Court, Appellate Division: Safer v. Estate of Pack. Atl Report 677: 1188-93, 1996.11648314
Offit K, Groeger E, Turner S, et al.: The "duty to warn" a patient's family members about hereditary disease risks. JAMA 292 (12): 1469-73, 2004.15383518
Storm C, Agarwal R, Offit K: Ethical and legal implications of cancer genetic testing: do physicians have a duty to warn patients' relatives about possible genetic risks? J Oncol Pract 4 (5): 229-30, 2008.20856700
Offit K, Thom P: Ethicolegal aspects of cancer genetics. Cancer Treat Res 155: 1-14, 2010.20517685
Suter S: Legal Challenges in Genetics, Including Duty to Warn and Genetic Discrimination. Cold Spring Harb Perspect Med 10 (4): , 2020.31548231
Rothstein MA: Reconsidering the duty to warn genetically at-risk relatives. Genet Med 20 (3): 285-290, 2018.29388945
Dheensa S, Fenwick A, Shkedi-Rafid S, et al.: Health-care professionals' responsibility to patients' relatives in genetic medicine: a systematic review and synthesis of empirical research. Genet Med 18 (4): 290-301, 2016.26110233
Meggiolaro N, Barlow-Stewart K, Dunlop K, et al.: Disclosure to genetic relatives without consent - Australian genetic professionals' awareness of the health privacy law. BMC Med Ethics 21 (1): 13, 2020.32019532
Mitchell C, Ploem C, Chico V, et al.: Exploring the potential duty of care in clinical genomics under UK law. Med Law Int 17 (3): 158-182, 2017.28943725
d'Audiffret Van Haecke D, de Montgolfier S: Genetic diseases and information to relatives: practical and ethical issues for professionals after introduction of a legal framework in France. Eur J Hum Genet 26 (6): 786-795, 2018.29487415
U.S. Department of Health & Human Services: Health Information Privacy: Health Information of Deceased Individuals. Washington, DC: U.S. Department of Health & Human Services, 2013. Available online (https://www.hhs.gov/hipaa/for-professionals/privacy/guidance/health-information-of-deceased-individuals/index.html). Last accessed December 9, 2024.
Health Insurance Portability and Accountability Act of 1996, Public Law 104-191, 104th Congress. Washington, DC: 1996. Also available online (https://www.gpo.gov/fdsys/pkg/PLAW-104publ191/pdf/PLAW-104publ191.pdf). Last accessed December 9, 2024.
US Department of Health and Human Services: OCR Privacy Brief: Summary of the HIPAA Privacy Rule. Washington, DC: US Department of Health and Human Services, 2002. Also available online (https://www.hhs.gov/sites/default/files/privacysummary.pdf). Last accessed December 9, 2024.
Evans BJ, Jarvik GP: Impact of HIPAA's minimum necessary standard on genomic data sharing. Genet Med 20 (5): 531-535, 2018.28914268
Amendola LM, Horike-Pyne M, Trinidad SB, et al.: Patients' Choices for Return of Exome Sequencing Results to Relatives in the Event of Their Death. J Law Med Ethics 43 (3): 476-85, 2015.26479557
Daniels M, Wathoo C, Brusco L, et al.: Active Disclosure of Secondary Germline Findings to Deceased Research Participants' Personal Representatives: Process and Outcomes. JCO Precis Oncol 1: , 2017.31552380
Chan B, Facio FM, Eidem H, et al.: Genomic inheritances: disclosing individual research results from whole-exome sequencing to deceased participants' relatives. Am J Bioeth 12 (10): 1-8, 2012.22974017
Gordon DR, Radecki Breitkopf C, Robinson M, et al.: Should Researchers Offer Results to Family Members of Cancer Biobank Participants? A Mixed-Methods Study of Proband and Family Preferences. AJOB Empir Bioeth 10 (1): 1-22, 2019 Jan-Mar.30596322
Wolf SM, Scholtes E, Koenig BA, et al.: Pragmatic Tools for Sharing Genomic Research Results with the Relatives of Living and Deceased Research Participants. J Law Med Ethics 46 (1): 87-109, 2018.30008546
Gatter K: Informed Consent for Genetic Testing in Autopsy. Arch Pathol Lab Med 144 (6): 674-676, 2020.31986078
Elger BS, Michaud K, Fellmann F, et al.: Sudden death: ethical and legal problems of post-mortem forensic genetic testing for hereditary cardiac diseases. Clin Genet 77 (3): 287-92, 2010.19863545
Wolf SM, Branum R, Koenig BA, et al.: Returning a Research Participant's Genomic Results to Relatives: Analysis and Recommendations. J Law Med Ethics 43 (3): 440-63, 2015.26479555
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 2.2024. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed September 18, 2024.
Meinhardt RA: HHS proposes HIPAA privacy rule changes. Provider 28 (6): 37-8, 41, 2002.12068487
Koplin JJ, Savulescu J, Vears DF: Why genomics researchers are sometimes morally required to hunt for secondary findings. BMC Med Ethics 21 (1): 11, 2020.32005225
Miller DT, Lee K, Chung WK, et al.: ACMG SF v3.0 list for reporting of secondary findings in clinical exome and genome sequencing: a policy statement of the American College of Medical Genetics and Genomics (ACMG). Genet Med 23 (8): 1381-1390, 2021.34012068
Miller DT, Lee K, Chung WK, et al.: Correction to: ACMG SF v3.0 list for reporting of secondary findings in clinical exome and genome sequencing: a policy statement of the American College of Medical Genetics and Genomics (ACMG). Genet Med 23 (8): 1582-1584, 2021.34345026
Miller DT, Lee K, Gordon AS, et al.: Recommendations for reporting of secondary findings in clinical exome and genome sequencing, 2021 update: a policy statement of the American College of Medical Genetics and Genomics (ACMG). Genet Med 23 (8): 1391-1398, 2021.34012069
Green RC, Berg JS, Grody WW, et al.: ACMG recommendations for reporting of incidental findings in clinical exome and genome sequencing. Genet Med 15 (7): 565-74, 2013.23788249
ACMG Board of Directors: The use of ACMG secondary findings recommendations for general population screening: a policy statement of the American College of Medical Genetics and Genomics (ACMG). Genet Med 21 (7): 1467-1468, 2019.31019278
ACMG Board of Directors: Points to consider for informed consent for genome/exome sequencing. Genet Med 15 (9): 748-9, 2013.23970068
American College of Medical Genetics and Genomics: Incidental findings in clinical genomics: a clarification. Genet Med 15 (8): 664-6, 2013.23828017
Wiesner GL, Kulchak Rahm A, Appelbaum P, et al.: Returning Results in the Genomic Era: Initial Experiences of the eMERGE Network. J Pers Med 10 (2): , 2020.32349224
Schwartz MLB, McCormick CZ, Lazzeri AL, et al.: A Model for Genome-First Care: Returning Secondary Genomic Findings to Participants and Their Healthcare Providers in a Large Research Cohort. Am J Hum Genet 103 (3): 328-337, 2018.30100086
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Colorectal. Version 1.2023. Plymouth Meeting, PA: National Comprehensive Cancer Network, 2023. Available with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_colon.pdf) Last accessed June 28, 2023.
Bunnik EM, Janssens AC, Schermer MH: A tiered-layered-staged model for informed consent in personal genome testing. Eur J Hum Genet 21 (6): 596-601, 2013.23169494
Berg JS, Khoury MJ, Evans JP: Deploying whole genome sequencing in clinical practice and public health: meeting the challenge one bin at a time. Genet Med 13 (6): 499-504, 2011.21558861
Bombard Y, Robson M, Offit K: Revealing the incidentalome when targeting the tumor genome. JAMA 310 (8): 795-6, 2013.23982363
Dumbrava EI, Brusco L, Daniels M, et al.: Expanded analysis of secondary germline findings from matched tumor/normal sequencing identifies additional clinically significant mutations. JCO Precis Oncol 3: , 2019.31517177
Seifert BA, O'Daniel JM, Amin K, et al.: Germline Analysis from Tumor-Germline Sequencing Dyads to Identify Clinically Actionable Secondary Findings. Clin Cancer Res 22 (16): 4087-4094, 2016.27083775
Schrader KA, Cheng DT, Joseph V, et al.: Germline Variants in Targeted Tumor Sequencing Using Matched Normal DNA. JAMA Oncol 2 (1): 104-11, 2016.26556299
Hampel H: Genetic counseling and cascade genetic testing in Lynch syndrome. Fam Cancer 15 (3): 423-7, 2016.26969309
Bellcross CA, Bedrosian SR, Daniels E, et al.: Implementing screening for Lynch syndrome among patients with newly diagnosed colorectal cancer: summary of a public health/clinical collaborative meeting. Genet Med 14 (1): 152-62, 2012.22237445
Hampel H, Pearlman R, Beightol M, et al.: Assessment of Tumor Sequencing as a Replacement for Lynch Syndrome Screening and Current Molecular Tests for Patients With Colorectal Cancer. JAMA Oncol 4 (6): 806-813, 2018.29596542
Hampel H: Population Screening for Hereditary Colorectal Cancer. Surg Oncol Clin N Am 27 (2): 319-325, 2018.29496092
Manne SL, Meropol NJ, Weinberg DS, et al.: Facilitating informed decisions regarding microsatellite instability testing among high-risk individuals diagnosed with colorectal cancer. J Clin Oncol 28 (8): 1366-72, 2010.20142594
Beamer LC, Grant ML, Espenschied CR, et al.: Reflex immunohistochemistry and microsatellite instability testing of colorectal tumors for Lynch syndrome among US cancer programs and follow-up of abnormal results. J Clin Oncol 30 (10): 1058-63, 2012.22355048
Best M, Butow P, Jacobs C, et al.: Advanced cancer patient preferences for receiving molecular profiling results. Psychooncology 29 (10): 1533-1539, 2020.32544291
Wauters A, Van Hoyweghen I: Global trends on fears and concerns of genetic discrimination: a systematic literature review. J Hum Genet 61 (4): 275-82, 2016.26740237
Prince AE, Roche MI: Genetic information, non-discrimination, and privacy protections in genetic counseling practice. J Genet Couns 23 (6): 891-902, 2014.25063358
Parkman AA, Foland J, Anderson B, et al.: Public awareness of genetic nondiscrimination laws in four states and perceived importance of life insurance protections. J Genet Couns 24 (3): 512-21, 2015.25242499
Green RC, Lautenbach D, McGuire AL: GINA, genetic discrimination, and genomic medicine. N Engl J Med 372 (5): 397-9, 2015.25629736
Sankar P: Genetic privacy. Annu Rev Med 54: 393-407, 2003.12525680
Lowrey KM: Legal and ethical issues in cancer genetics nursing. Semin Oncol Nurs 20 (3): 203-8, 2004.15491030
Leib JR, Hoodfar E, Haidle JL, et al.: The new genetic privacy law: how GINA will affect patients seeking counseling and testing for inherited cancer risk. Community Oncology 5 (6): 351-4, 2008.
National Human Genome Research Institute: Genetic Discrimination. Bethesda, Md: National Human Genome Research Institute, 2020. Available online (https://www.genome.gov/about-genomics/policy-issues/Genetic-Discrimination). Last accessed December 9, 2024.
FORCE: Facing Our Risk of Cancer Empowered: Patient Protection and Affordable Care Act (PPACA). Tampa, Fla: FORCE: Facing Our Risk of Cancer Empowered, 2018. Available online (https://www.facingourrisk.org/understanding-brca-and-hboc/information/privacy-and-legal/affordable-care-act/). Last accessed December 9, 2024.
Asmonga D: Getting to know GINA. An overview of the Genetic Information Nondiscrimination Act. J AHIMA 79 (7): 18, 20, 22, 2008.18672722
National Human Genome Research Institute: "GINA": The Genetic Information Nondiscrimination Act of 2008: Information for Researchers and Health Care Professionals. Bethesda, MD: National Human Genome Research Institute, 2009. Available online (https://www.genome.gov/Pages/PolicyEthics/GeneticDiscrimination/GINAInfoDoc.pdf). Last accessed January 17, 2024.
United States Department of Labor: Frequently Asked Questions Regarding the Genetic Information Nondiscrimination Act. Washington, DC: United States Department of Labor, 2010. Available online (https://www.dol.gov/sites/default/files/ebsa/about-ebsa/our-activities/resource-center/faqs/gina.pdf). Last accessed January 17, 2024.
U.S. Equal Employment Opportunity Commission: The Genetic Information Nondiscrimination Act of 2008. Washington, DC: U.S. Equal Employment Opportunity Commission, 2008. Available online (https://www.eeoc.gov/laws/statutes/gina.cfm). Last accessed December 9, 2024.
Steck MB: Response to "Workplace Wellness Programs: Educating Patients and Families About Discrimination Via Disclosure of Genetic Information". Clin J Oncol Nurs 23 (2): 124, 2019.30880805
Hudson KL, Holohan MK, Collins FS: Keeping pace with the times--the Genetic Information Nondiscrimination Act of 2008. N Engl J Med 358 (25): 2661-3, 2008.18565857
Baruch S, Hudson K: Civilian and military genetics: nondiscrimination policy in a post-GINA world. Am J Hum Genet 83 (4): 435-44, 2008.18940308
Department of Defense: Office of the Secretary of Defense: Direct-to-Consumer Genetic Testing Advisory for Military Members: DOD memo on DNA testing. Washington, DC: Department of Defense, 2019. Available online (https://www.scribd.com/document/440727436/DOD-memo-on-DNA-testing). Last accessed January 17, 2024.

## Latest Updates to This Summary (01/03/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Genetic Testing

Added Desai et al. as reference 59.

Added Kilbride et al. as reference 61.

Added Jiang et al. as reference 85.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about cancer genetics risk assessment and counseling. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Cancer Genetics Risk Assessment and Counseling are:

- Kathleen A. Calzone, PhD, RN, AGN-BC, FAAN (National Cancer Institute)
- Suzanne C. O'Neill, PhD (Georgetown University)
- John M. Quillin, PhD, MPH, MS (Virginia Commonwealth University)
- Charite Ricker, MS, CGC (University of Southern California)
- Catharine Wang, PhD, MSc (Boston University School of Public Health)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ Cancer Genetics Risk Assessment and Counseling. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/risk-assessment-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389258]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).